# Melanoma Treatment (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of melanoma. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decision.

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## General Information About Melanoma

Melanoma is a malignant tumor of melanocytes, which are the cells that make the pigment melanin and are derived from the neural crest. Although most melanomas arise in the skin, they may also arise from mucosal surfaces or at other sites to which neural crest cells migrate, including the uveal tract. Uveal melanomas differ significantly from cutaneous melanoma in incidence, prognostic factors, molecular characteristics, and treatment. For more information, visit Intraocular (Uveal) Melanoma Treatment.

### Incidence and Mortality

Estimated new cases and deaths from melanoma in the United States in 2025:[1]

- New cases: 104,960.
- Deaths: 8,430.

Skin cancer is the most common malignancy diagnosed in the United States. Invasive melanoma represents about 1% of skin cancers but results in the most deaths.[1,2] Since the early 2000s, the incidence of melanoma in people younger than 50 years has declined by about 1% per year in men and stabilized in women. In people aged 50 years and older, the incidence has stabilized in men and increased by about 3% per year in women.[1] Older men are at highest risk of melanoma; however, it is the most common cancer in young adults aged 25 to 29 years and the second most common cancer in those aged 15 to 29 years.[3] Ocular melanoma is the most common cancer of the eye, with approximately 2,000 cases diagnosed annually.

### Risk Factors

Risk factors for melanoma include both intrinsic (genetic and phenotype) and extrinsic (environmental or exposure) factors:

- Sun exposure.
- Pigmentary characteristics.
- Multiple nevi.
- Family and personal history of melanoma.
- Immunosuppression.
- Environmental exposures.

For more information about risk factors, visit Skin Cancer Prevention and Genetics of Skin Cancer.

### Anatomy

Figure 1. Schematic representation of normal skin. Melanocytes are also present in normal skin and serve as the source cell for melanoma. The relatively avascular epidermis houses both basal cell keratinocytes and squamous epithelial keratinocytes, the source cells for basal cell carcinoma and squamous cell carcinoma, respectively. The separation between epidermis and dermis occurs at the basement membrane zone, located just inferior to the basal cell keratinocytes.

Schematic representation of normal skin; drawing shows normal skin anatomy, including the epidermis, dermis, hair follicles, sweat glands, hair shafts, veins, arteries, fatty tissue, nerves, lymph vessels, oil glands, and subcutaneous tissue. The pullout shows a close-up of the squamous cell and basal cell layers of the epidermis, the basement membrane in between the epidermis and dermis, and the dermis with blood vessels. Melanin is shown in the cells. A melanocyte is shown in the layer of basal cells at the deepest part of the epidermis.

### Screening

For more information, visit Skin Cancer Screening.

### Clinical Features

Melanoma occurs predominantly in adults, and more than 50% of the cases arise in apparently normal areas of the skin. Melanoma can occur anywhere, including on mucosal surfaces and the uvea. However, in women it occurs more commonly on the extremities, and in men it occurs most commonly on the trunk or head and neck.[4]

Early signs in a nevus that would suggest a malignant change include:

- Darker or variable discoloration.
- Itching.
- An increase in size or the development of satellite lesions.
- Ulceration or bleeding (later signs).

A common acronym used by medical professionals and the lay public to identify the suspicious features of pigmented lesions that may reflect malignant change is ABCDE:[5]

- Asymmetry of the lesion.
- Border irregularity.
- Color variation.
- Diameter >6 mm.
- Evolution or change in the lesion.

Figure 2. Melanomas with characteristic asymmetry, border irregularity, color variation, and large diameter.

Photographs showing a large, asymmetrical, red and brown lesion on the skin (panel 1); a brown lesion with a large and irregular border on the skin (panel 2); and a large, asymmetrical, scaly, red and brown lesion on the skin (panel 3).

### Diagnosis

A biopsy, preferably by local excision, should be performed for any suspicious lesions. Suspicious lesions should never be shaved off or cauterized. An experienced pathologist should examine the specimens to allow for microstaging.

Studies show that distinguishing between benign pigmented lesions and early melanomas can be difficult, and even experienced dermatopathologists can have differing opinions. To reduce the possibility of misdiagnosis for an individual patient, a second review by an independent qualified pathologist should be considered.[6,7] Agreement between pathologists in the histological diagnosis of melanomas and benign pigmented lesions has been found to be considerably variable.[6,7]

Evidence (discordance in histological evaluation):

1. One study found that there was discordance in the diagnosis of melanoma versus benign lesions in 37 of 140 cases examined by a panel of experienced dermatopathologists. For the histological classification of cutaneous melanoma, the highest concordance was attained for Breslow thickness and presence of ulceration, while the agreement was poor for other histological features such as Clark level of invasion, presence of regression, and lymphocytic infiltration.[6]
2. In another study, 38% of cases examined by a panel of expert pathologists had two or more discordant interpretations.[7]

### Prognostic Factors

Prognosis is affected by the characteristics of primary and metastatic tumors. The most important prognostic factors have been incorporated into the 2017 eighth edition of the American Joint Committee on Cancer (AJCC) staging manual and include:[4,8-10]

- Thickness and/or level of invasion of the melanoma.
- Ulceration or bleeding at the primary site.
- Number of regional lymph nodes involved, with distinction of clinically occult and clinically apparent.
- Presence of non-nodal regional disease, including microsatellites, satellites, and in-transit cutaneous or subcutaneous metastases.
- Systemic metastasis.
  - Site—nonvisceral versus lung versus all other visceral sites versus central nervous system.
  - Elevated serum lactate dehydrogenase level.

Patients who are younger, female, and who have melanomas on their extremities generally have better prognoses.[4,8,9,11]

The risk of relapse decreases substantially over time, although late relapses do occur.[12- 15] Long-term follow-up is important for detection of recurrence, managing long-term effects, and surveillance of new lesions.

### Related Subtypes

Mucosal melanoma arises from melanocytes within the mucosal lining of the respiratory, gastrointestinal, or genitourinary tracts. This is a rare subgroup, representing only 1.4% of melanomas.[16] The etiology of mucosal melanomas remains unclear, but whole-genome sequencing reveals mutational signatures unrelated to UV radiation, which is distinct from cutaneous melanomas.[17] Diagnosis is often delayed due to the location of these lesions, a lack of symptoms, and potential amelanotic appearance.[18] There is no clear consensus on staging definitions for mucosal melanoma, and the AJCC eighth edition TNM (tumor, node, metastasis) staging is only used for head and neck mucosal melanomas.[10] The overall prognosis is poor and varies by location.

### References

American Cancer Society: Cancer Facts and Figures 2025. American Cancer Society, 2025. Available online (https://www.cancer.org/content/dam/cancer-org/research/cancer-facts-and-statistics/annual-cancer-facts-and-figures/2025/2025-cancer-facts-and-figures-acs.pdf). Last accessed January 16, 2025.
Melanoma. Bethesda, Md: National Library of Medicine, 2012. Available online (https://medlineplus.gov/melanoma.html). Last accessed May 1, 2025.
Bleyer A, O’Leary M, Barr R, et al., eds.: Cancer Epidemiology in Older Adolescents and Young Adults 15 to 29 Years of Age, Including SEER Incidence and Survival: 1975-2000. National Cancer Institute, 2006. NIH Pub. No. 06-5767. Available online (https://seer.cancer.gov/archive/publications/aya/). Last accessed May 1, 2025.
Slingluff CI Jr, Flaherty K, Rosenberg SA, et al.: Cutaneous melanoma. In: DeVita VT Jr, Lawrence TS, Rosenberg SA: Cancer: Principles and Practice of Oncology. 9th ed. Lippincott Williams & Wilkins, 2011, pp 1643-91.
Abbasi NR, Shaw HM, Rigel DS, et al.: Early diagnosis of cutaneous melanoma: revisiting the ABCD criteria. JAMA 292 (22): 2771-6, 2004.15585738
Corona R, Mele A, Amini M, et al.: Interobserver variability on the histopathologic diagnosis of cutaneous melanoma and other pigmented skin lesions. J Clin Oncol 14 (4): 1218-23, 1996.8648377 96243085
Farmer ER, Gonin R, Hanna MP: Discordance in the histopathologic diagnosis of melanoma and melanocytic nevi between expert pathologists. Hum Pathol 27 (6): 528-31, 1996.8666360 96251214
Balch CM, Soong S, Ross MI, et al.: Long-term results of a multi-institutional randomized trial comparing prognostic factors and surgical results for intermediate thickness melanomas (1.0 to 4.0 mm). Intergroup Melanoma Surgical Trial. Ann Surg Oncol 7 (2): 87-97, 2000.10761786 20222423
Manola J, Atkins M, Ibrahim J, et al.: Prognostic factors in metastatic melanoma: a pooled analysis of Eastern Cooperative Oncology Group trials. J Clin Oncol 18 (22): 3782-93, 2000.11078491 20530733
Melanoma of the Skin. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp. 563–85.
Balch CM, Gershenwald JE, Soong SJ, et al.: Final version of 2009 AJCC melanoma staging and classification. J Clin Oncol 27 (36): 6199-206, 2009.19917835
Shen P, Guenther JM, Wanek LA, et al.: Can elective lymph node dissection decrease the frequency and mortality rate of late melanoma recurrences? Ann Surg Oncol 7 (2): 114-9, 2000.10761789 20222426
Tsao H, Cosimi AB, Sober AJ: Ultra-late recurrence (15 years or longer) of cutaneous melanoma. Cancer 79 (12): 2361-70, 1997.9191524 97334858
Sarac E, Wilhelmi J, Thomas I, et al.: Late recurrence of melanoma after 10 years - Is the course of the disease different from early recurrences? J Eur Acad Dermatol Venereol 34 (5): 977-983, 2020.31758713
Faries MB, Steen S, Ye X, et al.: Late recurrence in melanoma: clinical implications of lost dormancy. J Am Coll Surg 217 (1): 27-34; discussion 34-6, 2013.23643694
McLaughlin CC, Wu XC, Jemal A, et al.: Incidence of noncutaneous melanomas in the U.S. Cancer 103 (5): 1000-7, 2005.15651058
Hayward NK, Wilmott JS, Waddell N, et al.: Whole-genome landscapes of major melanoma subtypes. Nature 545 (7653): 175-180, 2017.28467829
Thomas NE, Kricker A, Waxweiler WT, et al.: Comparison of clinicopathologic features and survival of histopathologically amelanotic and pigmented melanomas: a population-based study. JAMA Dermatol 150 (12): 1306-314, 2014.25162299

## Cellular and Molecular Classification of Melanoma

The descriptive terms for clinicopathological cellular subtypes of malignant melanoma are of historical interest only; they do not have independent prognostic or therapeutic significance. These cellular subtypes include:

- Superficial spreading.
- Nodular.
- Lentigo maligna.
- Acral lentiginous (palmar/plantar and subungual).
- Miscellaneous unusual types:
  - Mucosal lentiginous (oral and genital).
  - Desmoplastic.
  - Verrucous.

### Genomic Classification

#### Cutaneous melanoma

The Cancer Genome Atlas (TCGA) Network performed an integrative multiplatform characterization of 333 cutaneous melanomas from 331 patients.[1] Using six types of molecular analysis at the DNA, RNA, and protein levels, the researchers identified four major genomic subtypes:

- BRAF-altered.
- RAS-altered.
- NF1-altered.
- Triple wild-type.

Genomic subtypes may suggest drug targets and clinical trial design, as well as guide clinical decision-making for targeted therapies. For more information, visit Table 1.

Targeted therapies have demonstrated efficacy and received U.S. Food and Drug Administration approval for the BRAF-altered subtype of melanoma. Combination therapies with a BRAF plus a MEK inhibitor have shown improvement in outcomes over a single-agent inhibitor alone. However, virtually all patients acquire resistance to this therapy and experience disease relapse. Therefore, clinical trials remain an important option for patients with melanoma and a BRAF pathogenic variant and other genomic subtypes of melanoma. For more information, visit the individual treatment sections.

A variety of immunotherapies have been approved for the treatment of melanoma regardless of genetic subtype. The benefit of immunotherapy has not been associated with a specific pathogenic variant or molecular subtype. The TCGA analysis identified immune markers (in a subset within each molecular subtype) that were associated with improved survival and that may have implications for immunotherapy. Identification of predictive biomarkers remains an active area of research. For more information, visit the individual treatment sections.

Table 1. Multiplatform Analysis: Pathogenic Variant, Copy Number, Whole Genome, miRNA/RNA Expression, Protein Expression in Cutaneous Melanoma^a^

Genomic Subtype | % Samples With Pathogenic Variant | Increased Lymphocytic Infiltration (%) | Clinical Management Implications for Targeted Therapy^b,c^
| | | FDA Approved | | Research^d^ (single agent or in combination)
BRAF-altered | 52 | ~ 30 | BRAF inhibitors^e^ | | CDK inhibitors, PI3K/Akt/mTOR inhibitors, ERK inhibitors, IDH1 inhibitors, EZH2 inhibitors, Aurora kinase inhibitors, ARID2 chromatin remodelers
| | | – Vemurafenib | | CDK inhibitors, PI3K/Akt/mTOR inhibitors, ERK inhibitors, IDH1 inhibitors, EZH2 inhibitors, Aurora kinase inhibitors, ARID2 chromatin remodelers
| | | –Dabrafenib | | CDK inhibitors, PI3K/Akt/mTOR inhibitors, ERK inhibitors, IDH1 inhibitors, EZH2 inhibitors, Aurora kinase inhibitors, ARID2 chromatin remodelers
| | | –Encorafenib | | CDK inhibitors, PI3K/Akt/mTOR inhibitors, ERK inhibitors, IDH1 inhibitors, EZH2 inhibitors, Aurora kinase inhibitors, ARID2 chromatin remodelers
| | | MEK inhibitors | | CDK inhibitors, PI3K/Akt/mTOR inhibitors, ERK inhibitors, IDH1 inhibitors, EZH2 inhibitors, Aurora kinase inhibitors, ARID2 chromatin remodelers
| | | –Trametinib | | CDK inhibitors, PI3K/Akt/mTOR inhibitors, ERK inhibitors, IDH1 inhibitors, EZH2 inhibitors, Aurora kinase inhibitors, ARID2 chromatin remodelers
| | | –Cobimetinib | | CDK inhibitors, PI3K/Akt/mTOR inhibitors, ERK inhibitors, IDH1 inhibitors, EZH2 inhibitors, Aurora kinase inhibitors, ARID2 chromatin remodelers
| | | –Binimetinib | | CDK inhibitors, PI3K/Akt/mTOR inhibitors, ERK inhibitors, IDH1 inhibitors, EZH2 inhibitors, Aurora kinase inhibitors, ARID2 chromatin remodelers
| | | Combination of BRAF + MEK inhibitors | | CDK inhibitors, PI3K/Akt/mTOR inhibitors, ERK inhibitors, IDH1 inhibitors, EZH2 inhibitors, Aurora kinase inhibitors, ARID2 chromatin remodelers
| | | –Vemurafenib + cobimetinib | | CDK inhibitors, PI3K/Akt/mTOR inhibitors, ERK inhibitors, IDH1 inhibitors, EZH2 inhibitors, Aurora kinase inhibitors, ARID2 chromatin remodelers
| | | –Dabrafenib + trametinib | | CDK inhibitors, PI3K/Akt/mTOR inhibitors, ERK inhibitors, IDH1 inhibitors, EZH2 inhibitors, Aurora kinase inhibitors, ARID2 chromatin remodelers
| | | –Encorafenib + binimetinib | | CDK inhibitors, PI3K/Akt/mTOR inhibitors, ERK inhibitors, IDH1 inhibitors, EZH2 inhibitors, Aurora kinase inhibitors, ARID2 chromatin remodelers
RAS-altered (NRAS, HRAS, and KRAS ) | 28 | ~ 25 | | | MEK inhibitors, CDK inhibitors, PI3K/Akt/mTOR inhibitors, ERK inhibitors, IDH1 inhibitors, EZH2 inhibitors, Aurora kinase inhibitors, ARID2 chromatin remodelers
NF1-altered | 14 | ~ 25 | | | PI3K/Akt/mTOR inhibitors, ERK inhibitors, IDH1 inhibitors, EZH2 inhibitors, ARID2 chromatin remodelers
Triple WT^f^ | 14.5 | ~ 40 | | | KIT-altered/amplified CDK inhibitors (i.e., imatinib and dasatinib), MDM2/p53 interaction inhibitors, PI3K/Akt/mTOR inhibitors, IDH1 inhibitors, EZH2 inhibitors

FDA = U.S. Food and Drug Administration; WT = wild-type.

^a^Primary melanoma with matched normal samples; N = 67 (20%). Metastatic melanoma with matched normal samples; N = 266 (80%). Matched is defined as sample from the same patient.

^b^The indications for immunotherapy are not known to be determined or limited by genomic subtype.

^c^Risks and benefits of single versus combination therapies are detailed in the Treatment Option Overview for Melanoma section of this summary.

^d^Research includes but is not limited to these examples. Clinical trials (https://www.cancer.gov/research/participate/clinical-trials) are posted on clinicaltrials.gov.

^e^Indicated when variant is diagnosed by an FDA-approved assay.

^f^Triple WT was defined as a heterogeneous subgroup lacking BRAF, NRAS, HRAS, and KRAS, and NF1 pathogenic variants.

#### Uveal melanoma

Uveal melanomas differ significantly from cutaneous melanomas. ln one series, 83% of 186 uveal melanomas were found to have a constitutively active somatic pathogenic variant in GNAQ or GNA11.[2,3] For more information, visit Intraocular (Uveal) Melanoma Treatment.

### References

Cancer Genome Atlas Network: Genomic Classification of Cutaneous Melanoma. Cell 161 (7): 1681-96, 2015.26091043
Van Raamsdonk CD, Bezrookove V, Green G, et al.: Frequent somatic mutations of GNAQ in uveal melanoma and blue naevi. Nature 457 (7229): 599-602, 2009.19078957
Van Raamsdonk CD, Griewank KG, Crosby MB, et al.: Mutations in GNA11 in uveal melanoma. N Engl J Med 363 (23): 2191-9, 2010.21083380

## Stage Information for Melanoma

Clinical staging is based on the thickness and ulceration status of the primary tumor, and whether the tumor has spread to regional lymph nodes or distant sites. For melanoma that is clinically confined to the primary site, the chance of lymph node or systemic metastases increases as the thickness and depth of local invasion increases, which worsens the prognosis. Melanoma can spread by local extension (through lymphatics) and/or by hematogenous routes to distant sites. Any organ may be involved by metastases, but the lungs and liver are common sites.

The microstage of malignant melanoma is determined on histological examination by the vertical thickness of the lesion in millimeters (Breslow classification) and/or the anatomical level of local invasion (Clark classification). The Breslow thickness is more reproducible and more accurately predicts subsequent behavior of malignant melanoma in lesions thicker than 1.5 mm and should always be reported.

Accurate microstaging of the primary tumor requires careful histological evaluation of the entire specimen by an experienced pathologist.

### Clark Classification (Level of Invasion)

Table 2. Clark Classification (Level of Invasion)

Level of Invasion | Description
Level I | Lesions involving only the epidermis (in situ melanoma); not an invasive lesion.
Level II | Invasion of the papillary dermis; does not reach the papillary-reticular dermal interface.
Level III | Invasion fills and expands the papillary dermis but does not penetrate the reticular dermis.
Level IV | Invasion into the reticular dermis but not into the subcutaneous tissue.
Level V | Invasion through the reticular dermis into the subcutaneous tissue.

### AJCC Stage Groupings and TNM Definitions

The American Joint Committee on Cancer (AJCC) has designated staging by TNM (tumor, node, metastasis) classification to define melanoma.[1]

Cancers staged using this staging system include cutaneous melanoma. Cancers not staged using this system include melanoma of the conjunctiva; melanoma of the uvea; mucosal melanoma arising in the head and neck; mucosal melanoma of the urethra, vagina, rectum, and anus; Merkel cell carcinoma; and squamous cell carcinoma.[1]

AJCC Prognostic Stage Groups-Clinical (cTNM)

Table 3. Definition of cTNM Stage 0^a^

Stage | TNM | T Category (Thickness/Ulceration Status) | N Category (No. of Tumor-Involved Regional Lymph Nodes/Presence of In-Transit, Satellite, and/or Microsatellite Metastases) | M Category (Anatomic Site/LDH Level)
0 | Tis, N0, M0 | Tis = Melanoma in situ.^b^ | N0 = No regional metastases detected. | M0 = No evidence of distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis; c = clinical; LDH = lactate dehydrogenase; No. = number.

^a^Adapted from AJCC: Melanoma of the Skin. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 563–85.

^b^Thickness and ulceration status not applicable.

Table 4. Definition of cTNM Stages IA and IB^a^

Stage | TNM | T Category (Thickness/Ulceration Status) | N Category (No. of Tumor-Involved Regional Lymph Nodes/Presence of In-Transit, Satellite, and/or Microsatellite Metastases) | M Category (Anatomic Site/LDH Level)
IA | T1a, N0, M0 | T1a = <0.8 mm/without ulceration. | N0 = No regional metastases detected. | M0 = No evidence of distant metastasis.
IB | T1b, N0, M0 | T1b = <0.8 mm with ulceration; 0.8–1.0 mm with or without ulceration. | N0 = No regional metastases detected. | M0 = No evidence of distant metastasis.
IB | T2a, N0, M0 | T2a = >1.0–2.0 mm/without ulceration. | N0 = No regional metastases detected. | M0 = No evidence of distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis; c = clinical; LDH = lactate dehydrogenase; No. = number.

^a^Adapted from AJCC: Melanoma of the Skin. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 563–85.

Table 5. Definition of cTNM Stages IIA, IIB, and IIC^a^

Stage | TNM | T Category (Thickness/Ulceration Status) | N Category (No. of Tumor-Involved Regional Lymph Nodes/Presence of In-Transit, Satellite, and/or Microsatellite Metastases) | M Category (Anatomic Site/LDH Level)
IIA | T2b, N0, M0 | T2b = >1.0–2.0 mm/with ulceration. | N0 = No regional metastases detected. | M0 = No evidence of distant metastasis.
IIA | T3a, N0, M0 | T3a = >2.0–4.0 mm/without ulceration. | N0 = No regional metastases detected. | M0 = No evidence of distant metastasis.
IIB | T3b, N0, M0 | T3b = >2.0–4.0 mm/with ulceration. | N0 = No regional metastases detected. | M0 = No evidence of distant metastasis.
IIB | T4a, N0, M0 | T4a = >4.0 mm/without ulceration. | N0 = No regional metastases detected. | M0 = No evidence of distant metastasis.
IIC | T4b, N0, M0 | T4b = >4.0 mm/with ulceration. | N0 = No regional metastases detected. | M0 = No evidence of distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis; c = clinical; LDH = lactate dehydrogenase; No. = number.

^a^Adapted from AJCC: Melanoma of the Skin. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 563–85.

Table 6. Definition of cTNM Stage III^a^

Stage | TNM | T Category (Thickness/Ulceration Status) | N Category (No. of Tumor-Involved Regional Lymph Nodes/Presence of In-Transit, Satellite, and/or Microsatellite Metastases) | M Category (Anatomic Site/LDH)
III | Any T, Tis, ≥N1, M0 | TX = Primary tumor cannot be assessed.^b,d^ | N1a = One clinically occult node^e ^/in-transit, satellite, and/or microsatellite metastases not present. | M0 = No evidence of distant metastasis.
III | Any T, Tis, ≥N1, M0 | T0 = No evidence of primary tumor.^c,d^ | N1a = One clinically occult node^e ^/in-transit, satellite, and/or microsatellite metastases not present. | M0 = No evidence of distant metastasis.
III | Any T, Tis, ≥N1, M0 | Tis = Melanoma in situ.^d^ | N1b = One clinically detected node/in-transit, satellite, and/or microsatellite metastases not present. | M0 = No evidence of distant metastasis.
III | Any T, Tis, ≥N1, M0 | T1a = <0.8 mm/without ulceration. | N1c = No regional lymph node disease/in-transit, satellite, and/or microsatellite metastases present. | M0 = No evidence of distant metastasis.
III | Any T, Tis, ≥N1, M0 | T1b = <0.8 mm with ulceration; 0.8–1.0 mm with or without ulceration. | N2a = Two or three clinically occult nodes^e^/in-transit, satellite, and/or microsatellite metastases not present. | M0 = No evidence of distant metastasis.
III | Any T, Tis, ≥N1, M0 | T2a = >1.0–2.0 mm/without ulceration. | N2b = Two or three nodes at least one of which was clinically detected/in-transit, satellite, and or microsatellite metastases not present. | M0 = No evidence of distant metastasis.
III | Any T, Tis, ≥N1, M0 | T2b = >1.0–2.0 mm/with ulceration. | N2c = One clinically occult or clinically detected node/in-transit, satellite, and/or microsatellite metastases present. | M0 = No evidence of distant metastasis.
III | Any T, Tis, ≥N1, M0 | T3a = >2.0–4.0 mm/without ulceration. | N3a = Four or more clinically occult nodes^e^/in-transit, satellite, and/or microsatellite metastases not present. | M0 = No evidence of distant metastasis.
III | Any T, Tis, ≥N1, M0 | T3b = >2.0–4.0 mm/with ulceration. | N3b = Four or more nodes, at least one of which was clinically detected, or presence of any number of matted nodes/in-transit, satellite, and/or microsatellite metastases not present. | M0 = No evidence of distant metastasis.
III | Any T, Tis, ≥N1, M0 | T4a = >4.0 mm/without ulceration. | N3c = Two or more clinically occult or clinically detected nodes and/or presence of any number of matted nodes/in-transit, satellite, and/or microsatellite metastases present. | M0 = No evidence of distant metastasis.
III | Any T, Tis, ≥N1, M0 | T4b = >4.0 mm/with ulceration. | N3c = Two or more clinically occult or clinically detected nodes and/or presence of any number of matted nodes/in-transit, satellite, and/or microsatellite metastases present. | M0 = No evidence of distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis; c = clinical; LDH = lactate dehydrogenase; No. = number.

^a^Adapted from AJCC: Melanoma of the Skin. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 563–85.

^b^For example, diagnosis by curettage.

^c^For example, unknown primary or completely regressed melanoma.

^d^Thickness and ulceration status not applicable.

^e^Detected by sentinel lymph node biopsy.

Table 7. Definition of cTNM Stage IV^a^

Stage | TNM | T Category (Thickness/Ulceration Status) | N Category (No. of Tumor-Involved Regional Lymph Nodes/Presence of In-Transit, Satellite, and/or Microsatellite Metastases) | M Category (Anatomic Site/LDH Level)
IV | Any T, Any N, M1 | Any T = Visit Table 6 for description. | NX = Regional nodes not assessed;^b^ N0 = No regional metastases; ≥N1 = Visit Table 6 for description. | M1 = Evidence of distant metastasis.
IV | Any T, Any N, M1 | Any T = Visit Table 6 for description. | NX = Regional nodes not assessed;^b^ N0 = No regional metastases; ≥N1 = Visit Table 6 for description. | –M1a = Distant metastasis to skin, soft tissue including muscle, and/or nonregional lymph nodes [M1a(0) = LDH not elevated; M1a(1) = LDH elevated].
IV | Any T, Any N, M1 | Any T = Visit Table 6 for description. | NX = Regional nodes not assessed;^b^ N0 = No regional metastases; ≥N1 = Visit Table 6 for description. | –M1b = Distant metastasis to lung with or without M1a sites of disease [M1b(0) = LDH not elevated; M1b(1) = LDH elevated].
IV | Any T, Any N, M1 | Any T = Visit Table 6 for description. | NX = Regional nodes not assessed;^b^ N0 = No regional metastases; ≥N1 = Visit Table 6 for description. | –M1c = Distant metastasis to non-CNS visceral sites with or without M1a or M1b sites of disease [M1c(0) = LDH not elevated; OR M1c(1) = LDH elevated].
IV | Any T, Any N, M1 | Any T = Visit Table 6 for description. | NX = Regional nodes not assessed;^b^ N0 = No regional metastases; ≥N1 = Visit Table 6 for description. | –M1d = Distant metastasis to CNS with or without M1a, M1b, or M1c sites of disease [M1d(0) = LDH not elevated; M1d(1) = LDH elevated].

T = primary tumor; N = regional lymph node; M = distant metastasis; c = clinical; CNS = central nervous system; LDH = lactate dehydrogenase; No. = number.

^a^Adapted from AJCC: Melanoma of the Skin. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 563–85.

^b^For example, sentinel lymph node biopsy not performed, regional nodes previously removed for another reason. (Exception: pathological N category is not required for T1 melanomas, use cN).

AJCC Prognostic Stage Groups-Pathological (pTNM)

Table 8. Definition of pTNM Stage 0^a,b^

Stage | TNM | T Category (Thickness/Ulceration Status) | N Category (No. of Tumor-Involved Regional Lymph Nodes/Presence of In-Transit, Satellite, and/or Microsatellite Metastases) | M Category (Anatomic Site/LDH Level) | Illustration
0 | Tis, N0, M0 | Tis = Melanoma in situ.^b,c^ | N0 = No regional metastases detected. | M0 = No evidence of distant metastasis. | Stage 0 melanoma; drawing shows an abnormal area on the surface of the skin and abnormal melanocytes in the epidermis (outer layer of the skin). Also shown are the dermis (inner layer of the skin) and the subcutaneous tissue below the dermis.

T = primary tumor; N = regional lymph node; M = distant metastasis; cN = clinical N; LDH = lactate dehydrogenase; No. = number; p = pathological.

^a^Adapted from AJCC: Melanoma of the Skin. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 563–85.

^b^Pathological stage 0 (melanoma in situ) and T1 do not require pathological evaluation of lymph nodes to complete pathological staging; use cN information to assign their pathological stage.

^c^Thickness and ulceration status not applicable.

Table 9. Definition of pTNM Stages IA and IB^a,b^

Stage | TNM | T Category (Thickness/Ulceration Status) | N Category (No. of Tumor-Involved Regional Lymph Nodes/Presence of In-Transit, Satellite, and/or Microsatellite Metastases) | M Category (Anatomic Site/LDH Level) | Illustration
IA | T1a, N0, M0 | T1a = <0.8 mm/without ulceration. | N0 = No regional metastases detected. | M0 = No evidence of distant metastasis. | Two-panel drawing of stage I melanoma; the panel on the left shows a stage IA tumor that is not more than 1 millimeter thick, with ulceration (a break in the skin) and without ulceration. The panel on the right shows a stage IB tumor that is more than 1 but not more than 2 millimeters thick, without ulceration. Also shown are the epidermis (outer layer of the skin), the dermis (inner layer of the skin), and the subcutaneous tissue below the dermis.
IA | T1b, N0, M0 | T1b = <0.8 mm with ulceration; 0.8–1.0 mm with or without ulceration. | N0 = No regional metastases detected. | M0 = No evidence of distant metastasis.
IB | T2a, N0, M0 | T2a = >1.0–2.0 mm/without ulceration. | N0 = No regional metastases detected. | M0 = No evidence of distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis; cN = clinical N; LDH = lactate dehydrogenase; No. = number; p = pathological.

^a^Adapted from AJCC: Melanoma of the Skin. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 563–85.

^b^Pathological stage 0 (melanoma in situ) and T1 do not require pathological evaluation of lymph nodes to complete pathological staging; use cN information to assign their pathological stage.

Table 10. Definition of pTNM Stages IIA, IIB, and IIC^a^

Stage | TNM | T Category (Thickness/Ulceration Status) | N Category (No. of Tumor-Involved Regional Lymph Nodes/Presence of In-Transit, Satellite, and/or Microsatellite Metastases) | M Category (Anatomic Site/LDH Level) | Illustration
IIA | T2b, N0, M0 | T2b = >1.0–2.0 mm/with ulceration. | N0 = No regional metastases detected. | M0 = No evidence of distant metastasis. | Two-panel drawing of stage IIA melanoma; the panel on the left shows a tumor that is more than 1 but not more than 2 millimeters thick, with ulceration (a break in the skin). The panel on the right shows a tumor that is more than 2 but not more than 4 millimeters thick, without ulceration. Also shown are the epidermis (outer layer of the skin), the dermis (inner layer of the skin), and the subcutaneous tissue below the dermis.
IIA | T3a, N0, M0 | T3a = >2.0–4.0 mm/without ulceration. | N0 = No regional metastases detected. | M0 = No evidence of distant metastasis.
IIB | T3b, N0, M0 | T3b = >2.0–4.0 mm/with ulceration. | N0 = No regional metastases detected. | M0 = No evidence of distant metastasis. | Two-panel drawing of stage IIB melanoma; the panel on the left shows a tumor that is more than 2 but not more than 4 millimeters thick, with ulceration (a break in the skin). There is also an inset that shows 2 millimeters is about the size of a new crayon point and 5 millimeters is about the size of a pencil-top eraser. The panel on the right shows a tumor that is more than 4 millimeters thick, without ulceration. There is also an inset that shows 5 millimeters is about the size of a pencil-top eraser. Also shown are the epidermis (outer layer of the skin), the dermis (inner layer of the skin), and the subcutaneous tissue below the dermis.
IIB | T4a, N0, M0 | T4a = >4.0 mm/without ulceration. | N0 = No regional metastases detected. | M0 = No evidence of distant metastasis.
IIC | T4b, N0, M0 | T4b = >4.0 mm/with ulceration. | N0 = No regional metastases detected. | M0 = No evidence of distant metastasis. | Stage IIC melanoma; drawing shows a tumor that is more than 4 millimeters thick, with ulceration (a break in the skin). Also shown are the epidermis (outer layer of the skin), the dermis (inner layer of the skin), and the subcutaneous tissue below the dermis.

T = primary tumor; N = regional lymph node; M = distant metastasis; LDH = lactate dehydrogenase; No. = number; p = pathological.

^a^Adapted from AJCC: Melanoma of the Skin. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 563–85.

Table 11. Definition of pTNM Stages IIIA, IIIB, IIIC, and IIID^a^

Stage | TNM | T Category (Thickness/Ulceration Status) | N Category (No. of Tumor-Involved Regional Lymph Nodes/Presence of In-Transit, Satellite, and/or Microsatellite Metastases) | M Category (Anatomic Site/LDH Level)
IIIA | T1a/b–T2a, N1a or N2a, M0 | T1a = <0.8 mm/without ulceration/T1b = <0.8 mm with ulceration; 0.8–1.0 mm with or without ulceration. | N1a = One clinically occult node^b^/in-transit, satellite, and/or microsatellite metastases not present; OR N2a = Two or three clinically occult nodes^b^/in-transit, satellite, and/or microsatellite metastases not present. | M0 = No evidence of distant metastasis.
IIIA | T1a/b–T2a, N1a or N2a, M0 | T2a = >1.0–2.0 mm/without ulceration. | | M0 = No evidence of distant metastasis.
IIIB | T0, N1b, N1c, M0 | T0 = No evidence of primary tumor.^c,d^ | N1b = One clinically detected node/in-transit, satellite, and/or microsatellite metastases not present. | M0 = No evidence of distant metastasis.
IIIB | T0, N1b, N1c, M0 | T0 = No evidence of primary tumor.^c,d^ | N1c = No regional lymph node disease/in-transit, satellite, and/or microsatellite metastases present. | M0 = No evidence of distant metastasis.
IIIB | T1a/b–T2a, N1b/c or N2b, M0 | T1a = <0.8 mm/without ulceration/T1b <0.8 mm with ulceration; 0.8–1.0 mm with or without ulceration. | N1b = One clinically detected node/in-transit, satellite, and/or microsatellite metastases not present;/N1c = No regional lymph node disease/in-transit, satellite, and/or microsatellite metastases present; OR | M0 = No evidence of distant metastasis.
IIIB | T1a/b–T2a, N1b/c or N2b, M0 | T2a = >1.0–2.0 mm/without ulceration. | | M0 = No evidence of distant metastasis.
IIIB | T1a/b–T2a, N1b/c or N2b, M0 | T2a = >1.0–2.0 mm/without ulceration. | N2b = Two or three nodes at least one of which was clinically detected/in-transit, satellite, and or microsatellite metastases not present. | M0 = No evidence of distant metastasis.
IIIB | T2b/T3a, N1a–N2b, M0 | T2b = >1.0–2.0 mm/with ulceration/T3a = >2.0–4.0 mm/without ulceration. | N1a = One clinically occult node^b^/in-transit, satellite, and/or microsatellite metastases not present. | M0 = No evidence of distant metastasis.
IIIB | T2b/T3a, N1a–N2b, M0 | T2b = >1.0–2.0 mm/with ulceration/T3a = >2.0–4.0 mm/without ulceration. | N1b = One clinically detected node/in-transit, satellite, and/or microsatellite metastases not present. | M0 = No evidence of distant metastasis.
IIIB | T2b/T3a, N1a–N2b, M0 | T2b = >1.0–2.0 mm/with ulceration/T3a = >2.0–4.0 mm/without ulceration. | N1c = No regional lymph node disease/in-transit, satellite, and/or microsatellite metastases present. | M0 = No evidence of distant metastasis.
IIIB | T2b/T3a, N1a–N2b, M0 | T2b = >1.0–2.0 mm/with ulceration/T3a = >2.0–4.0 mm/without ulceration. | N2a = Two or three clinically occult nodes^b^/in-transit, satellite, and/or microsatellite metastases not present. | M0 = No evidence of distant metastasis.
IIIB | T2b/T3a, N1a–N2b, M0 | T2b = >1.0–2.0 mm/with ulceration/T3a = >2.0–4.0 mm/without ulceration. | N2b = Two or three nodes, at least one of which was clinically detected/in-transit, satellite, and/or microsatellite metastases not present. | M0 = No evidence of distant metastasis.
IIIC | T0, N2b, N2c, N3b, or N3c, M0 | T0 = No evidence of primary tumor.^c,d^ | N2b = Two or three nodes, at least one of which was clinically detected/in-transit, satellite, and/or microsatellite metastases not present. | M0 = No evidence of distant metastasis.
IIIC | T0, N2b, N2c, N3b, or N3c, M0 | T0 = No evidence of primary tumor.^c,d^ | N2c = One clinically occult or clinically detected node/in-transit, satellite, and/or microsatellite metastases present. | M0 = No evidence of distant metastasis.
IIIC | T0, N2b, N2c, N3b, or N3c, M0 | T0 = No evidence of primary tumor.^c,d^ | N3b = Four or more nodes, at least one of which was clinically detected, or presence of any number of matted nodes/in-transit, satellite, and/or microsatellite metastases not present; OR | M0 = No evidence of distant metastasis.
IIIC | T0, N2b, N2c, N3b, or N3c, M0 | T0 = No evidence of primary tumor.^c,d^ | N3c = Two or more clinically occult or clinically detected nodes and/or presence of any number of matted nodes/in-transit, satellite, and/or microsatellite metastases present. | M0 = No evidence of distant metastasis.
IIIC | T1a–T3a, N2c or N3a/b/c, M0 | T1a = <0.8 mm/without ulceration/T1b = <0.8 mm with ulceration; 0.8–1.0 mm with or without ulceration. | N2c = One clinically occult or clinically detected node/in-transit, satellite, and/or microsatellite metastases present; OR | M0 = No evidence of distant metastasis.
IIIC | T1a–T3a, N2c or N3a/b/c, M0 | T2a = >1.0–2.0 mm/without ulceration. | N2c = One clinically occult or clinically detected node/in-transit, satellite, and/or microsatellite metastases present; OR | M0 = No evidence of distant metastasis.
IIIC | T1a–T3a, N2c or N3a/b/c, M0 | T2b = >1.0–2.0 mm/with ulceration. | N2c = One clinically occult or clinically detected node/in-transit, satellite, and/or microsatellite metastases present; OR | M0 = No evidence of distant metastasis.
IIIC | T1a–T3a, N2c or N3a/b/c, M0 | T2b = >1.0–2.0 mm/with ulceration. | N3a = Four or more clinically occult nodes^b^/in-transit, satellite, and/or microsatellite metastases not present. | M0 = No evidence of distant metastasis.
IIIC | T1a–T3a, N2c or N3a/b/c, M0 | T2b = >1.0–2.0 mm/with ulceration. | N3b = Four or more nodes, at least one of which was clinically detected, or presence of any number of matted nodes/in-transit, satellite, and/or microsatellite metastases not present. | M0 = No evidence of distant metastasis.
IIIC | T1a–T3a, N2c or N3a/b/c, M0 | T3a = >2.0–4.0 mm/without ulceration. | N3c = Two or more clinically occult or clinically detected nodes and/or presence of any number of matted nodes/in-transit, satellite, and/or microsatellite metastases present. | M0 = No evidence of distant metastasis.
IIIC | T3b/T4a, Any N ≥N1, M0 | T3b = >2.0–4.0 mm/with ulceration/T4a = >4.0 mm/without ulceration. | N1a = One clinically occult node^b^/in-transit, satellite, and/or microsatellite metastases not present. | M0 = No evidence of distant metastasis.
IIIC | T3b/T4a, Any N ≥N1, M0 | T3b = >2.0–4.0 mm/with ulceration/T4a = >4.0 mm/without ulceration. | N1b = One clinically detected node/in-transit, satellite, and/or microsatellite metastases not present. | M0 = No evidence of distant metastasis.
IIIC | T3b/T4a, Any N ≥N1, M0 | T3b = >2.0–4.0 mm/with ulceration/T4a = >4.0 mm/without ulceration. | N1c = No regional lymph node disease/in-transit, satellite, and/or microsatellite metastases present. | M0 = No evidence of distant metastasis.
IIIC | T3b/T4a, Any N ≥N1, M0 | T3b = >2.0–4.0 mm/with ulceration/T4a = >4.0 mm/without ulceration. | N2a = Two or three clinically occult nodes^b^/in-transit, satellite, and/or microsatellite metastases not present. | M0 = No evidence of distant metastasis.
IIIC | T3b/T4a, Any N ≥N1, M0 | T3b = >2.0–4.0 mm/with ulceration/T4a = >4.0 mm/without ulceration. | N2b = Two or three nodes, at least one of which was clinically detected/in-transit, satellite, and/or microsatellite metastases not present. | M0 = No evidence of distant metastasis.
IIIC | T3b/T4a, Any N ≥N1, M0 | T3b = >2.0–4.0 mm/with ulceration/T4a = >4.0 mm/without ulceration. | N2c = One clinically occult or clinically detected node/in-transit, satellite, and/or microsatellite metastases present. | M0 = No evidence of distant metastasis.
IIIC | T3b/T4a, Any N ≥N1, M0 | T3b = >2.0–4.0 mm/with ulceration/T4a = >4.0 mm/without ulceration. | N3a = Four or more clinically occult nodes^b^/in-transit, satellite, and/or microsatellite metastases not present. | M0 = No evidence of distant metastasis.
IIIC | T3b/T4a, Any N ≥N1, M0 | T3b = >2.0–4.0 mm/with ulceration/T4a = >4.0 mm/without ulceration. | N3b = Four or more nodes, at least one of which was clinically detected, or presence of any number of matted nodes/in-transit, satellite, and/or microsatellite metastases not present. | M0 = No evidence of distant metastasis.
IIIC | T3b/T4a, Any N ≥N1, M0 | T3b = >2.0–4.0 mm/with ulceration/T4a = >4.0 mm/without ulceration. | N3c = Two or more clinically occult or clinically detected nodes and/or presence of any number of matted nodes/in-transit, satellite, and/or microsatellite metastases present. | M0 = No evidence of distant metastasis.
IIIC | T4b, N1a–N2c, M0 | T4b = >4.0 mm/with ulceration. | N1a = One clinically occult node^b^/in-transit, satellite, and/or microsatellite metastases not present. | M0 = No evidence of distant metastasis.
IIIC | T4b, N1a–N2c, M0 | T4b = >4.0 mm/with ulceration. | N1b = One clinically detected node/in-transit, satellite, and/or microsatellite metastases not present. | M0 = No evidence of distant metastasis.
IIIC | T4b, N1a–N2c, M0 | T4b = >4.0 mm/with ulceration. | N1c = No regional lymph node disease/in-transit, satellite, and/or microsatellite metastases present. | M0 = No evidence of distant metastasis.
IIIC | T4b, N1a–N2c, M0 | T4b = >4.0 mm/with ulceration. | N2a = Two or three clinically occult nodes^b^/in-transit, satellite, and/or microsatellite metastases not present. | M0 = No evidence of distant metastasis.
IIIC | T4b, N1a–N2c, M0 | T4b = >4.0 mm/with ulceration. | N2b = Two or three nodes, at least one of which was clinically detected/in-transit, satellite, and/or microsatellite metastases not present. | M0 = No evidence of distant metastasis.
IIIC | T4b, N1a–N2c, M0 | T4b = >4.0 mm/with ulceration. | N2c = One clinically occult or clinically detected node/in-transit, satellite, and/or microsatellite metastases present. | M0 = No evidence of distant metastasis.
IIID | T4b, N3a/b/c, M0 | T4b = >4.0 mm/with ulceration. | N3a = Four or more clinically occult nodes^b^/in-transit, satellite, and/or microsatellite metastases not present. | M0 = No evidence of distant metastasis.
IIID | T4b, N3a/b/c, M0 | T4b = >4.0 mm/with ulceration. | N3b = Four or more nodes, at least one of which was clinically detected, or presence of any number of matted nodes/in-transit, satellite, and/or microsatellite metastases not present. | M0 = No evidence of distant metastasis.
IIID | T4b, N3a/b/c, M0 | T4b = >4.0 mm/with ulceration. | N3c = Two or more clinically occult or clinically detected nodes and/or presence of any number of matted nodes/in-transit, satellite, and/or microsatellite metastases present. | M0 = No evidence of distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis; LDH = lactate dehydrogenase; No. = number; p = pathological.

^a^Adapted from AJCC: Melanoma of the Skin. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 563–85.

^b^Detected by sentinel lymph node biopsy.

^c^For example, unknown primary or completely regressed melanoma.

^d^Thickness and ulceration status not applicable.

Table 12. Definition of pTNM Stage IV^a^

Stage | TNM | T Category (Thickness/Ulceration Status) | N Category (No. of Tumor-Involved Regional Lymph Nodes/Presence of In-Transit, Satellite, and/or Microsatellite Metastases) | M Category (Anatomic Site/LDH Level) | Illustration
IV | Any T, Tis, Any N, M1 | Any T = Visit Table 6 for description. | NX = Regional nodes not assessed;^d^ N0 = No regional metastases; ≥N1 = Visit Table 6 for description. | M1 = Evidence of distant metastasis. | Stage IV melanoma; drawing shows other parts of the body where melanoma may spread, including the brain, spinal cord, lung, liver, gastrointestinal (GI) tract, bone, muscle, and distant lymph nodes. An inset shows cancer cells spreading through the blood and lymph system to another part of the body where a metastatic tumor has formed.
IV | Any T, Tis, Any N, M1 | Tis = Melanoma in situ.^b,c^ | NX = Regional nodes not assessed;^d^ N0 = No regional metastases; ≥N1 = Visit Table 6 for description. | –M1a = Distant metastasis to skin, soft tissue including muscle, and/or nonregional lymph nodes [M1a(0) = LDH not elevated; M1a(1) = LDH elevated].
IV | Any T, Tis, Any N, M1 | Tis = Melanoma in situ.^b,c^ | NX = Regional nodes not assessed;^d^ N0 = No regional metastases; ≥N1 = Visit Table 6 for description. | –M1b = Distant metastasis to lung with or without M1a sites of disease [M1b(0) = LDH not elevated; M1b(1) = LDH elevated].
IV | Any T, Tis, Any N, M1 | Tis = Melanoma in situ.^b,c^ | NX = Regional nodes not assessed;^d^ N0 = No regional metastases; ≥N1 = Visit Table 6 for description. | –M1c - Distant metastasis to non-CNS visceral sites with or without M1a or M1b sites of disease [M1c(0) = LDH not elevated; M1c(1) = LDH elevated].
IV | Any T, Tis, Any N, M1 | Tis = Melanoma in situ.^b,c^ | NX = Regional nodes not assessed;^d^ N0 = No regional metastases; ≥N1 = Visit Table 6 for description. | –M1d = Distant metastasis to CNS with or without M1a, M1b, or M1c sites of disease [M1d(0) = LDH not elevated; M1d(1) = LDH elevated].

T = primary tumor; N = regional lymph node; M = distant metastasis; cN = clinical N; CNS = central nervous system; LDH = lactate dehydrogenase; No. = number; p = pathological.

^a^Adapted from AJCC: Melanoma of the Skin. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 563–85.

^b^For example, sentinel lymph node biopsy not performed, regional nodes previously removed for another reason. (Exception: pathological N category is not required for T1 melanomas, use cN).

^c^Pathological stage 0 (melanoma in situ) and T1 do not require pathological evaluation of lymph nodes to complete pathological staging; use cN information to assign their pathological stage.

^d^Thickness and ulceration status not applicable.

### References

Melanoma of the Skin. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp. 563–85.

## Treatment Option Overview for Melanoma

Table 13. Treatment Options for Melanoma

Stage (TNM Staging Criteria) | Treatment Options^a^
Stage 0 melanoma | Excision
Stage IA melanoma | Excision +/− sentinel lymph node biopsy
Stage IB melanoma | Excision with lymph node management
Stage II melanoma | Excision with lymph node management
Stage II melanoma | Adjuvant therapy
Resectable Stage III melanoma | Excision +/− lymph node management
Resectable Stage III melanoma | Neoadjuvant therapy
Resectable Stage III melanoma | Adjuvant therapy
Resectable Stage III melanoma | Combination immunotherapies, including vaccines (under clinical evaluation)
Resectable Stage III melanoma | Adjuvant therapies that target a known pathogenic variant, e.g., KIT (under clinical evaluation)
Resectable Stage III melanoma | Intralesional therapies (under clinical evaluation)
Unresectable Stage III, Stage IV, and Recurrent melanoma | Immunotherapy
Unresectable Stage III, Stage IV, and Recurrent melanoma | Signal transduction inhibitors
Unresectable Stage III, Stage IV, and Recurrent melanoma | Intralesional therapy
Unresectable Stage III, Stage IV, and Recurrent melanoma | Adjunctive local/regional therapy including surgical resection
Unresectable Stage III, Stage IV, and Recurrent melanoma | Palliative therapy
Unresectable Stage III, Stage IV, and Recurrent melanoma | Targeted therapy with single agents or combination therapy (under clinical evaluation)
Unresectable Stage III, Stage IV, and Recurrent melanoma | Combinations of immunotherapy and targeted therapy (under clinical evaluation)
Unresectable Stage III, Stage IV, and Recurrent melanoma | Intralesional injections (e.g., oncolytic viruses) (under clinical evaluation)
Unresectable Stage III, Stage IV, and Recurrent melanoma | Complete surgical resection of all known disease versus best medical therapy (under clinical evaluation)
Unresectable Stage III, Stage IV, and Recurrent melanoma | Isolated limb perfusion for unresectable extremity melanoma (under clinical evaluation)
Unresectable Stage III, Stage IV, and Recurrent melanoma | Systemic therapy for unresectable disease (under clinical evaluation)

^a^Clinical trials are an important option for patients with all stages of melanoma because advances in understanding the aberrant molecular and biological pathways have led to rapid drug development. Standard treatment options are available in many clinical trials. Information about ongoing clinical trials is available from the NCI website (https://www.cancer.gov/research/participate/clinical-trials).

### Excision

Surgical excision remains the primary modality for treating localized melanoma. Cutaneous melanomas that have not spread beyond the initial site are highly curable. Localized melanoma is excised with margins proportional to the microstage of the primary lesion.

Standardizing treatment for mucosal melanoma is difficult due to the paucity of prospective data in this rare subgroup. Surgery remains the cornerstone of therapy. Local excision is performed when feasible, as radical resection has not conferred a survival advantage in retrospective studies.[1-3] Optimal excision margins have not been prospectively studied, but the ultimate goal is to obtain negative histological margins.[4]

#### Lymph node management

##### Sentinel lymph node biopsy (SLNB)

Lymphatic mapping and SLNB should be considered to assess the presence of occult metastasis in the regional lymph nodes of patients with primary tumors measuring at least 0.8 mm thick with clinically negative nodes. These procedures may identify individuals who can avoid regional lymph node dissection and individuals who may benefit from adjuvant therapy.[5-10]

Multiple studies have demonstrated the diagnostic accuracy of SLNB, with false-negative rates of 0% to 2%.[5,10-15] To ensure accurate identification of the sentinel lymph node, lymphatic mapping and removal of the sentinel lymph node are ideally performed during the same operation as the wide excision of the primary melanoma.

If micrometastatic melanoma is detected, active surveillance with ultrasound of the draining nodal basin is an acceptable treatment recommendation that has widely replaced complete lymph node dissection (CLND). A complete regional lymphadenectomy can be considered in select populations.

For clinically node-negative patients, there is insufficient evidence to define the role of SLNB in sinonasal, anorectal, or vaginal melanoma. However, SLNB has shown feasibility and accuracy in vulvar melanoma.[16,17] Therapeutic dissection is indicated for clinically positive regional nodes in the absence of distant disease.

##### Complete lymph node dissection (CLND)

Patients can consider CLND for regional control if the sentinel node(s) is microscopically or macroscopically positive.

### Adjuvant Therapy

Adjuvant therapy options for patients at high risk of recurrence after complete resection include checkpoint inhibitors and combination signal transduction inhibitor therapy. Ipilimumab was the first checkpoint inhibitor to be approved by the U.S. Food and Drug Administration (FDA) as adjuvant therapy. It has demonstrated improved overall survival (OS) when given at 10 mg/kg (ipi10), compared with placebo (EORTC 18071 (https://www.cancer.gov/clinicaltrials/NCT00636168) [NCT00636168]).[18] However, ipi10 has significant toxicity at this dose. The North American Intergroup Trial E1609 (https://www.cancer.gov/clinicaltrials/NCT01274338) (NCT01274338), designed with three treatment groups, compared ipi10 with ipilimumab at a lower dose of 3 mg/kg (ipi3) (approved for metastatic melanoma) and with high-dose interferon (HDI). Patients who received ipi3 had a significant improvement in OS compared with ipi10.[19] These data do not support HDI as an adjuvant treatment option for melanoma.

Large randomized trials with nivolumab and pembrolizumab and with combination signal transduction inhibitors (dabrafenib plus trametinib) have shown a clinically significant impact on relapse-free survival (RFS). CheckMate 238 (https://www.cancer.gov/clinicaltrials/NCT02388906) (NCT02388906) compared nivolumab with ipi10 and found that nivolumab produced superior RFS and had a more tolerable safety profile.[20] Pembrolizumab produced superior RFS compared with placebo, with data on OS still maturing in the MK-3475-054/KEYNOTE-054 (https://www.cancer.gov/clinicaltrials/NCT02362594) trial (NCT02362594).[21] Dabrafenib plus trametinib produced superior RFS compared with placebo, with data on OS still maturing in the COMBI-AD (https://www.cancer.gov/clinicaltrials/NCT01682083) trial (NCT01682083).[22] Single-agent BRAF-inhibitor therapy with vemurafenib did not show improved RFS compared with placebo in the BRIM8 (https://www.cancer.gov/clinicaltrials/NCT01667419) trial (NCT01667419).[23]

The benefit of immunotherapy with ipilimumab, nivolumab, and pembrolizumab has been seen regardless of programmed death-ligand 1 (PD-L1) expression or the presence of BRAF pathogenic variants. Combination signal transduction inhibitor therapy is an additional option for patients with BRAF variants.

Participation in clinical trials designed to identify treatments that will further extend RFS and OS with less toxicity and shorter treatment schedules is an important option for all patients.

### Neoadjuvant Therapy

Neoadjuvant pembrolizumab can be considered for patients with high-risk node-positive disease or resectable metastatic disease based on the results of a phase II trial (SWOG S1801 (https://www.cancer.gov/clinicaltrials/NCT03698019) [NCT03698019]). In the trial, patients who received 1 year of neoadjuvant and adjuvant pembrolizumab had improved event-free survival (EFS) compared with those who underwent primary resection and received adjuvant pembrolizumab.[24] A total of 313 patients with resectable macroscopic stage IIIB to stage IV melanoma were randomly assigned to receive either (1) three cycles of neoadjuvant pembrolizumab (200 mg intravenously [IV] every 3 weeks) followed by surgery and fifteen cycles of adjuvant pembrolizumab or (2) primary surgery followed by eighteen cycles of adjuvant pembrolizumab (200 mg IV every 3 weeks).

At a median follow-up of 15 months, the EFS rate was 72% in patients who received neoadjuvant immunotherapy and 49% in patients who received adjuvant therapy. Neoadjuvant pembrolizumab did not significantly increase toxicity in the perioperative period compared with adjuvant therapy. OS data are not available yet. The FDA has not approved this regimen, pending the completion of a randomized phase III trial.

### Systematic Treatment for Unresectable Stage III, Stage IV, and Recurrent Disease

Treatment options for patients with metastatic melanoma have rapidly expanded over the last decade. Two approaches—checkpoint inhibition and targeting the mitogen-activated protein kinase pathway—have improved OS in randomized trials. Given the rapid development of new agents and combinations, patients may consider a clinical trial for initial treatment and at the time of any subsequent progression.

#### Immunotherapy

##### Checkpoint inhibitors

Pembrolizumab, nivolumab, ipilimumab, and relatlimab (in a fixed-dose formulation with nivolumab) are checkpoint inhibitors approved by the FDA. Each has demonstrated the ability to impact OS against different comparators in unresectable or advanced disease. Multiple phase III trials are in progress to determine the optimal sequencing of immunotherapies, immunotherapy with targeted therapy, and whether combinations of immunotherapies or immunotherapy plus targeted therapy are superior for increasing OS.

##### Interleukin-2 (IL-2)

The FDA approved IL-2 in 1998 because of durable complete response rates in a minority of patients (6%–7%) with previously treated metastatic melanoma in eight phase I and II studies. Phase III trials have not been conducted to compare high-dose IL-2 with other treatments or to determine the impact on OS.

##### Dual checkpoint inhibition

The combination of an anti–programmed death-1 (PD-1) antibody and an anti–cytotoxic T-lymphocyte antigen-4 (CTLA-4) antibody (nivolumab and ipilimumab) has prolonged progression-free survival (PFS) and OS compared with ipilimumab monotherapy. However, this combination is associated with significant toxicity.

Studies have demonstrated a PFS benefit for patients who receive the combination of nivolumab and the anti–lymphocyte-activation gene-3 (LAG-3) antibody relatlimab, compared with nivolumab monotherapy.[25] OS and response rate data are immature.

#### Signal transduction inhibitors

Studies indicate that both BRAF and MEK inhibitors can significantly impact the natural history of melanoma, although they do not appear to be curative as single agents. Three combination regimens of BRAF and MEK inhibitors have improved PFS and OS compared with BRAF inhibitor monotherapy.

##### BRAF inhibitors

###### Vemurafenib

Vemurafenib, approved by the FDA in 2011, has improved PFS and OS in patients with unresectable or advanced disease. Vemurafenib is an orally available, small-molecule, selective BRAF V600E kinase inhibitor, and its indication is limited to patients with a demonstrated BRAF V600E pathogenic variant by an FDA-approved test.[15]

###### Dabrafenib

Dabrafenib is an orally available, small-molecule, selective BRAF inhibitor that was approved by the FDA in 2013. An international multicenter trial (BREAK-3 (https://www.cancer.gov/clinicaltrials/NCT01227889) [NCT01227889]) showed that dabrafenib improved PFS when compared with dacarbazine.[26]

###### Encorafenib

Encorafenib is an orally available, small-molecule, selective BRAF inhibitor. The FDA approved encorafenib in 2018 in combination with the MEK inhibitor binimetinib. A phase III randomized study demonstrated that encorafenib improved PFS and OS when compared with vemurafenib monotherapy.[27]

##### MEK inhibitors

###### Trametinib

Trametinib is an orally available, small-molecule, selective inhibitor of MEK1 and MEK2. The FDA approved trametinib in 2013 for patients with unresectable or metastatic melanoma with BRAF V600E or V600K pathogenic variants. Trametinib demonstrated improved PFS when compared with dacarbazine.[28]

###### Cobimetinib

Cobimetinib is an orally available, small-molecule, selective MEK inhibitor. The FDA approved cobimetinib in 2015 for use in combination with the BRAF inhibitor vemurafenib. For more information, visit the Combination signal transduction inhibitor therapy section.

###### Binimetinib

Binimetinib is an orally available, small-molecule, selective MEK1 and MEK2 inhibitor. The FDA approved binimetinib in 2018 for use in combination with the BRAF inhibitor encorafenib.

##### c-KIT inhibitors

Early data suggest that mucosal or acral melanomas with activating pathogenic variants or amplifications in KIT may be sensitive to a variety of c-KIT inhibitors.[29-31] Phase II and phase III trials are available for patients with unresectable stage III or stage IV melanoma and a KIT pathogenic variant.

##### Combination signal transduction inhibitor therapy

The FDA approved the combination regimens dabrafenib plus trametinib, vemurafenib plus cobimetinib, and encorafenib plus binimetinib in patients with unresectable or metastatic melanomas that carry BRAF V600E or V600K pathogenic variants as confirmed by an FDA-approved test. The approvals were based on improved PFS and OS when compared with a single-agent BRAF inhibitor (either dabrafenib or vemurafenib).

##### Combination signal transduction inhibitor therapy plus anti–PD-L1 therapy

The triplet regimen of cobimetinib (MEK inhibitor), vemurafenib (BRAF kinase inhibitor), and atezolizumab (PD-L1 inhibitor) is an FDA-approved regimen. A phase III study showed improved PFS over the combination of cobimetinib and vemurafenib.[32] However, there was not a significant difference in OS between the arms of the study and there was a higher rate of toxicities in the combination arm. As such, this regimen is not commonly used.

#### Chemotherapy

##### Dacarbazine

Dacarbazine was approved in 1970 based on overall response rates. Phase III trials indicated an overall response rate of 10% to 20%, with rare complete responses observed. An impact on OS has not been demonstrated in randomized trials.[33-36] When used as a control arm for registration trials of ipilimumab and vemurafenib in previously untreated patients with metastatic melanoma, dacarbazine was shown to be inferior for OS.

##### Temozolomide

Temozolomide, an oral alkylating agent, appeared to be similar to IV dacarbazine in a randomized phase III trial with a primary end point of OS. However, because the trial was designed to demonstrate the superiority of temozolomide, which was not achieved, the trial was left with a sample size that was inadequate to provide statistical proof of noninferiority.[34]

#### Palliative local therapy

Regional lymphadenectomy may be used as palliative care for melanoma that is metastatic to distant, lymph node–bearing areas. Resection may be used as palliative care for isolated metastases to the lung, gastrointestinal tract, bone, or sometimes the brain, with occasional long-term survival.[20,37,38]

### References

Moreno MA, Roberts DB, Kupferman ME, et al.: Mucosal melanoma of the nose and paranasal sinuses, a contemporary experience from the M. D. Anderson Cancer Center. Cancer 116 (9): 2215-23, 2010.20198705
Iddings DM, Fleisig AJ, Chen SL, et al.: Practice patterns and outcomes for anorectal melanoma in the USA, reviewing three decades of treatment: is more extensive surgical resection beneficial in all patients? Ann Surg Oncol 17 (1): 40-4, 2010.19774417
Sugiyama VE, Chan JK, Shin JY, et al.: Vulvar melanoma: a multivariable analysis of 644 patients. Obstet Gynecol 110 (2 Pt 1): 296-301, 2007.17666603
Nilsson PJ, Ragnarsson-Olding BK: Importance of clear resection margins in anorectal malignant melanoma. Br J Surg 97 (1): 98-103, 2010.20013935
Shen P, Wanek LA, Morton DL: Is adjuvant radiotherapy necessary after positive lymph node dissection in head and neck melanomas? Ann Surg Oncol 7 (8): 554-9; discussion 560-1, 2000.11005552 20458562
Hochwald SN, Coit DG: Role of elective lymph node dissection in melanoma. Semin Surg Oncol 14 (4): 276-82, 1998.9588720 98248134
Wagner JD, Gordon MS, Chuang TY, et al.: Current therapy of cutaneous melanoma. Plast Reconstr Surg 105 (5): 1774-99; quiz 1800-1, 2000.10809113 20267110
Cascinelli N, Morabito A, Santinami M, et al.: Immediate or delayed dissection of regional nodes in patients with melanoma of the trunk: a randomised trial. WHO Melanoma Programme. Lancet 351 (9105): 793-6, 1998.9519951 98178773
Koops HS, Vaglini M, Suciu S, et al.: Prophylactic isolated limb perfusion for localized, high-risk limb melanoma: results of a multicenter randomized phase III trial. European Organization for Research and Treatment of Cancer Malignant Melanoma Cooperative Group Protocol 18832, the World Health Organization Melanoma Program Trial 15, and the North American Perfusion Group Southwest Oncology Group-8593. J Clin Oncol 16 (9): 2906-12, 1998.9738557 98408937
Wong SL, Balch CM, Hurley P, et al.: Sentinel lymph node biopsy for melanoma: American Society of Clinical Oncology and Society of Surgical Oncology joint clinical practice guideline. J Clin Oncol 30 (23): 2912-8, 2012.22778321
Kirkwood JM, Strawderman MH, Ernstoff MS, et al.: Interferon alfa-2b adjuvant therapy of high-risk resected cutaneous melanoma: the Eastern Cooperative Oncology Group Trial EST 1684. J Clin Oncol 14 (1): 7-17, 1996.8558223 96140275
Kirkwood JM, Ibrahim JG, Sondak VK, et al.: High- and low-dose interferon alfa-2b in high-risk melanoma: first analysis of intergroup trial E1690/S9111/C9190. J Clin Oncol 18 (12): 2444-58, 2000.10856105 20314663
Eggermont AM, Suciu S, Santinami M, et al.: Adjuvant therapy with pegylated interferon alfa-2b versus observation alone in resected stage III melanoma: final results of EORTC 18991, a randomised phase III trial. Lancet 372 (9633): 117-26, 2008.18620949
Hancock BW, Wheatley K, Harris S, et al.: Adjuvant interferon in high-risk melanoma: the AIM HIGH Study--United Kingdom Coordinating Committee on Cancer Research randomized study of adjuvant low-dose extended-duration interferon Alfa-2a in high-risk resected malignant melanoma. J Clin Oncol 22 (1): 53-61, 2004.14665609
Chapman PB, Hauschild A, Robert C, et al.: Improved survival with vemurafenib in melanoma with BRAF V600E mutation. N Engl J Med 364 (26): 2507-16, 2011.21639808
Leitao MM, Cheng X, Hamilton AL, et al.: Gynecologic Cancer InterGroup (GCIG) consensus review for vulvovaginal melanomas. Int J Gynecol Cancer 24 (9 Suppl 3): S117-22, 2014.24987924
Trifirò G, Travaini LL, Sanvito F, et al.: Sentinel node detection by lymphoscintigraphy and sentinel lymph node biopsy in vulvar melanoma. Eur J Nucl Med Mol Imaging 37 (4): 736-41, 2010.20107788
Eggermont AM, Chiarion-Sileni V, Grob JJ, et al.: Prolonged Survival in Stage III Melanoma with Ipilimumab Adjuvant Therapy. N Engl J Med 375 (19): 1845-1855, 2016.27717298
Tarhini AA, Lee SJ, Hodi FS, et al.: Phase III Study of Adjuvant Ipilimumab (3 or 10 mg/kg) Versus High-Dose Interferon Alfa-2b for Resected High-Risk Melanoma: North American Intergroup E1609. J Clin Oncol 38 (6): 567-575, 2020.31880964
Leo F, Cagini L, Rocmans P, et al.: Lung metastases from melanoma: when is surgical treatment warranted? Br J Cancer 83 (5): 569-72, 2000.10944593 20403919
Eggermont AMM, Blank CU, Mandala M, et al.: Adjuvant Pembrolizumab versus Placebo in Resected Stage III Melanoma. N Engl J Med 378 (19): 1789-1801, 2018.29658430
Long GV, Hauschild A, Santinami M, et al.: Adjuvant Dabrafenib plus Trametinib in Stage III BRAF-Mutated Melanoma. N Engl J Med 377 (19): 1813-1823, 2017.28891408
Maio M, Lewis K, Demidov L, et al.: Adjuvant vemurafenib in resected, BRAFV600 mutation-positive melanoma (BRIM8): a randomised, double-blind, placebo-controlled, multicentre, phase 3 trial. Lancet Oncol 19 (4): 510-520, 2018.29477665
Patel SP, Othus M, Chen Y, et al.: Neoadjuvant-Adjuvant or Adjuvant-Only Pembrolizumab in Advanced Melanoma. N Engl J Med 388 (9): 813-823, 2023.36856617
Tawbi HA, Schadendorf D, Lipson EJ, et al.: Relatlimab and Nivolumab versus Nivolumab in Untreated Advanced Melanoma. N Engl J Med 386 (1): 24-34, 2022.34986285
Hauschild A, Grob JJ, Demidov LV, et al.: Dabrafenib in BRAF-mutated metastatic melanoma: a multicentre, open-label, phase 3 randomised controlled trial. Lancet 380 (9839): 358-65, 2012.22735384
Dummer R, Ascierto PA, Gogas HJ, et al.: Overall survival in patients with BRAF-mutant melanoma receiving encorafenib plus binimetinib versus vemurafenib or encorafenib (COLUMBUS): a multicentre, open-label, randomised, phase 3 trial. Lancet Oncol 19 (10): 1315-1327, 2018.30219628
Flaherty KT, Robert C, Hersey P, et al.: Improved survival with MEK inhibition in BRAF-mutated melanoma. N Engl J Med 367 (2): 107-14, 2012.22663011
Hodi FS, Friedlander P, Corless CL, et al.: Major response to imatinib mesylate in KIT-mutated melanoma. J Clin Oncol 26 (12): 2046-51, 2008.18421059
Guo J, Si L, Kong Y, et al.: Phase II, open-label, single-arm trial of imatinib mesylate in patients with metastatic melanoma harboring c-Kit mutation or amplification. J Clin Oncol 29 (21): 2904-9, 2011.21690468
Carvajal RD, Antonescu CR, Wolchok JD, et al.: KIT as a therapeutic target in metastatic melanoma. JAMA 305 (22): 2327-34, 2011.21642685
Gutzmer R, Stroyakovskiy D, Gogas H, et al.: Atezolizumab, vemurafenib, and cobimetinib as first-line treatment for unresectable advanced BRAFV600 mutation-positive melanoma (IMspire150): primary analysis of the randomised, double-blind, placebo-controlled, phase 3 trial. Lancet 395 (10240): 1835-1844, 2020.32534646
Chapman PB, Einhorn LH, Meyers ML, et al.: Phase III multicenter randomized trial of the Dartmouth regimen versus dacarbazine in patients with metastatic melanoma. J Clin Oncol 17 (9): 2745-51, 1999.10561349 20030078
Middleton MR, Grob JJ, Aaronson N, et al.: Randomized phase III study of temozolomide versus dacarbazine in the treatment of patients with advanced metastatic malignant melanoma. J Clin Oncol 18 (1): 158-66, 2000.10623706
Avril MF, Aamdal S, Grob JJ, et al.: Fotemustine compared with dacarbazine in patients with disseminated malignant melanoma: a phase III study. J Clin Oncol 22 (6): 1118-25, 2004.15020614
Robert C, Thomas L, Bondarenko I, et al.: Ipilimumab plus dacarbazine for previously untreated metastatic melanoma. N Engl J Med 364 (26): 2517-26, 2011.21639810
Ollila DW, Hsueh EC, Stern SL, et al.: Metastasectomy for recurrent stage IV melanoma. J Surg Oncol 71 (4): 209-13, 1999.10440757 99370120
Gutman H, Hess KR, Kokotsakis JA, et al.: Surgery for abdominal metastases of cutaneous melanoma. World J Surg 25 (6): 750-8, 2001.11376411 21270604

## Treatment of Stage 0 Melanoma

### Treatment Options for Stage 0 Melanoma

Treatment options for stage 0 melanoma include:

1. Excision.

#### Excision

There is no high-level evidence to guide the recommended excision margins for stage 0 (or in situ) melanoma. Consensus guidelines recommend margins of at least 5 mm for stage 0 melanoma, with a goal of achieving microscopically negative margins. However, 5 mm margins may be inadequate for some cases of in situ melanoma, and wider margins may be required.[1,2]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Kunishige JH, Doan L, Brodland DG, et al.: Comparison of surgical margins for lentigo maligna versus melanoma in situ. J Am Acad Dermatol 81 (1): 204-212, 2019.31014825
Ellison PM, Zitelli JA, Brodland DG: Mohs micrographic surgery for melanoma: A prospective multicenter study. J Am Acad Dermatol 81 (3): 767-774, 2019.31150700

## Treatment of Stage IA Melanoma

### Treatment Options for Stage IA Melanoma

Treatment options for stage IA (pT1a or pT1b) melanoma include:

1. Excision with or without sentinel lymph node biopsy (SLNB).

#### Excision

No randomized controlled trials have assessed only melanomas that are less than 1 mm thick. Evidence from randomized controlled clinical trials that included patients with melanomas of this size suggests that they may be adequately treated with radial excision margins of 1 cm.

Evidence (excision):

1. A randomized trial that compared narrow margins (1 cm) with wide margins (≥3 cm) in 612 patients with melanomas no thicker than 2 mm included 359 patients with melanomas measuring 1 mm or less.[1,2][Level of evidence A1]
  - No difference was observed between the two groups in the development of metastatic disease, disease-free survival (DFS), or overall survival (OS).
  - There were no local recurrences in patients with melanomas measuring 1 mm or less in either cohort.
2. A Swedish multicenter study included 989 patients with primary melanomas located on the trunk or extremities with a tumor thickness between 0.8 mm and 2 mm. Patients were randomly assigned to undergo wide excision with margins of 2 cm (n = 476) or 5 cm (n = 513).[3][Level of evidence A1]
  - With a median follow-up of 11 years, there was no statistically significant difference in OS between the two groups.
  - With a median follow-up of 8 years, there was no statistically significant difference in recurrence-free survival between the two groups.
  - The local recurrence rate was 1%, and there was no significant difference between the treatment arms.
3. A European, multicenter, randomized trial compared margins of 2 cm (n = 161) versus 5 cm (n = 165) in 326 patients with primary melanomas with a thickness of 2.1 mm or less. The study included 141 patients with melanomas measuring 1 mm or less. [3,4]Level of evidence A1]
  - There was no statistically significant difference in 10-year DFS or OS between the two groups.
  - Local recurrence occurred in one patient treated with a 2-cm margin and four patients treated with 5-cm margins.

##### Sentinel lymph node biopsy

Lymphatic mapping and SLNB for patients with high-risk, thin melanomas (≥0.8 mm) or ulcerated lesions measuring less than 0.8 mm may identify individuals with occult nodal disease. These procedures should be considered, particularly if other adverse prognostic features are present. Patients with clinically occult regional nodal metastases may benefit from ultrasound surveillance of regional lymph nodes and adjuvant therapy.[5-10]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Veronesi U, Cascinelli N: Narrow excision (1-cm margin). A safe procedure for thin cutaneous melanoma. Arch Surg 126 (4): 438-41, 1991.2009058 91181985
Veronesi U, Cascinelli N, Adamus J, et al.: Thin stage I primary cutaneous malignant melanoma. Comparison of excision with margins of 1 or 3 cm. N Engl J Med 318 (18): 1159-62, 1988.3079582 88202029
Cohn-Cedermark G, Rutqvist LE, Andersson R, et al.: Long term results of a randomized study by the Swedish Melanoma Study Group on 2-cm versus 5-cm resection margins for patients with cutaneous melanoma with a tumor thickness of 0.8-2.0 mm. Cancer 89 (7): 1495-501, 2000.11013363 20469241
Balch CM, Soong SJ, Smith T, et al.: Long-term results of a prospective surgical trial comparing 2 cm vs. 4 cm excision margins for 740 patients with 1-4 mm melanomas. Ann Surg Oncol 8 (2): 101-8, 2001.11258773 21156211
Essner R, Conforti A, Kelley MC, et al.: Efficacy of lymphatic mapping, sentinel lymphadenectomy, and selective complete lymph node dissection as a therapeutic procedure for early-stage melanoma. Ann Surg Oncol 6 (5): 442-9, 1999 Jul-Aug.10458681 99385863
Gershenwald JE, Thompson W, Mansfield PF, et al.: Multi-institutional melanoma lymphatic mapping experience: the prognostic value of sentinel lymph node status in 612 stage I or II melanoma patients. J Clin Oncol 17 (3): 976-83, 1999.10071292 99168850
Mraz-Gernhard S, Sagebiel RW, Kashani-Sabet M, et al.: Prediction of sentinel lymph node micrometastasis by histological features in primary cutaneous malignant melanoma. Arch Dermatol 134 (8): 983-7, 1998.9722728 98389952
Morton DL, Thompson JF, Cochran AJ, et al.: Sentinel-node biopsy or nodal observation in melanoma. N Engl J Med 355 (13): 1307-17, 2006.17005948
Faries MB, Thompson JF, Cochran AJ, et al.: Completion Dissection or Observation for Sentinel-Node Metastasis in Melanoma. N Engl J Med 376 (23): 2211-2222, 2017.28591523
Leiter U, Stadler R, Mauch C, et al.: Complete lymph node dissection versus no dissection in patients with sentinel lymph node biopsy positive melanoma (DeCOG-SLT): a multicentre, randomised, phase 3 trial. Lancet Oncol 17 (6): 757-767, 2016.27161539

## Treatment of Stage IB Melanoma

### Treatment Options for Stage IB Melanoma

Treatment options for stage IB (pT2a) melanoma include:

1. Excision with lymph node management.

#### Excision

No randomized controlled trials have compared 1-cm margins with 2-cm margins for melanomas measuring 2 mm or thinner. Evidence suggests that lesions no thicker than 2 mm may be treated conservatively with clinical radial excision margins of 1 cm to 2 cm. The decision to pursue a 1-cm versus a 2-cm margin should be based on patient and lesion factors, including functional and cosmetic limitations.

Evidence (excision):

1. A randomized trial compared narrow margins (1 cm) with wide margins (≥3 cm) in 612 patients with melanomas no thicker than 2 mm.[1,2][Level of evidence A1]
  - No difference was observed between the two groups in the development of metastatic disease, disease-free survival (DFS), or overall survival (OS).
  - The risk of recurrence was 2.7% in patients with melanomas thicker than 1 mm who underwent narrow margins excision. No local recurrences occurred in the wider margin cohort.
2. A Swedish multicenter study included 989 patients with primary melanomas located on the trunk or extremities with a tumor thickness between 0.8 mm and 2 mm. Patients were randomly assigned to undergo wide excision with margins of either 2 cm (n = 476) or 5 cm (n = 513).[3][Level of evidence A1]
  - With a median follow-up of 11 years, there was no statistically significant difference in OS between the two treatment groups.
  - With a median follow-up of 8 years, there was no statistically significant difference in recurrence-free survival between the two groups.
  - The local recurrence rate was 1%, and there was no significant difference between the treatment arms.
3. A European, multicenter, randomized trial compared margins of 2 cm (n = 161) versus 5 cm (n = 165) in 326 patients with primary melanomas with a thickness of 2.1 mm or less. The study included 141 patients with melanomas measuring 1 mm or less.[4][Level of evidence A1]
  - There was no statistically significant difference in 10-year DFS or OS between the two treatment groups.
  - Local recurrence occurred in one patient treated with a 2-cm margin and four patients treated with 5-cm margins.
4. The Intergroup Melanoma Surgical Trial compared radial excision margins of 2 cm versus 4 cm in patients with melanomas of 1 mm to 4 mm in thickness.[5][Level of evidence A1]
  - With a median follow-up of 10 years, there was no significant difference in OS, disease-specific survival, or local recurrence between the two treatment groups.
5. A single-center retrospective study included 2,131 patients with melanomas between 1 mm and 2 mm (pT2) in thickness. The study compared excision with histological margins of 8 mm versus 16 mm (corresponding to 1-cm versus 2-cm clinical margins).[6][Level of evidence C1]
  - There was no significant difference in 5-year melanoma-specific survival (P = .210) or 5-year DFS (P = .202) between the two groups.
  - On multivariate analysis, peripheral excision margins did not influence local or in-transit recurrence.
6. Another single-center retrospective study included 576 patients with melanomas of 1 mm to 2 mm (pT2) in thickness. The study compared excision with clinical margins of 1 cm versus 2 cm .[7][Level of evidence C2]
  - The local recurrence rate was significantly higher in the 1-cm margin group than in the 2-cm margin group (3.6% vs. 0.9%; P = .044) on univariate analysis, but the rate was no longer significantly different on multivariate analysis.
  - There was no difference in OS between the two groups.

##### Lymph node management

Elective regional lymph node dissection has no proven benefit for patients with stage I melanoma.[8]

Lymphatic mapping and sentinel lymph node biopsy (SLNB) for patients who have tumors of intermediate thickness may identify individuals with occult nodal disease. Patients with clinically occult regional nodal metastases may benefit from ultrasound surveillance of regional lymph nodes and adjuvant therapy.[9-14]

Evidence (SLNB versus observation):

1. The International Multicenter Selective Lymphadenectomy Trial (MSLT-1) included 1,269 patients with intermediate-thickness (defined as 1.2–3.5 mm in this study) primary melanomas. The primary end point was melanoma-specific survival.[15][Level of evidence A1]
  - At a median follow-up of 59.8 months, there was no melanoma-specific survival advantage for patients randomly assigned to undergo wide excision plus SLNB, followed by immediate completion lymphadenectomy for node positivity versus nodal observation and delayed lymphadenectomy for subsequent nodal recurrence.
  - This trial was not designed to detect a difference in the impact of lymphadenectomy in patients with microscopic lymph node involvement.

Evidence (completion lymphadenectomy vs. observation with serial ultrasound of draining nodal basin):

1. The Multicenter Selective Lymphadenectomy Trial II (MSLT-II (https://www.cancer.gov/clinicaltrials/NCT00297895) [NCT00297895]) included 1,934 patients with primary melanomas and a positive sentinel node(s). Patients were randomly assigned to undergo either completion lymphadenectomy (n = 967) or nodal observation with ultrasound (n = 967). The primary end point was melanoma-specific survival.[13][Level of evidence A1]
  - At a follow-up of 3 years, there was no melanoma-specific survival advantage for patients randomly assigned to undergo either completion lymphadenectomy versus nodal observation with ultrasound and delayed lymphadenectomy for subsequent nodal recurrence (86% [±1.3%] vs. 86% [±1.2%]; hazard ratio [HR], 1.08; 95% confidence interval [CI], 0.88–1.34; P = .42).
  - At 3 years, the rate of nodal recurrence was 69% lower in the dissection group than in the observation group, with regional nodal disease control rates of 92% (±1.0%) versus 77% (±1.5%), respectively (HR, 0.31; 95% CI, 0.24–0.41; P < .001).
  - With a median follow-up of 43 months, there was no significant difference in distant metastasis–free survival (DMFS) between the two groups (HR, 1.10; 95% CI, 0.92–1.31; P = .31).
  - Adverse events were more common among the surgical cohort. Specifically, lymphedema occurred in 24.1% of patients in the dissection group versus 6.3% of patients in the observation group (P < .0001).
  - A subgroup analysis did not identify any group (i.e., patients with >1 positive sentinel lymph node or a sentinel lymph node tumor >1 mm in diameter) that would benefit from a complete lymph node dissection.
2. The DeCOG-SLT (https://www.cancer.gov/clinicaltrials/NCT02434107) trial (NCT02434107) included 483 patients with primary melanoma and microscopically detected nodal metastases. Patients were randomly assigned to undergo either completion lymphadenectomy (n = 240) or observation (n = 233). The primary end point was DMFS.[14][Level of evidence B1]
  - At a median follow-up of 35.5 months, there was no difference in DMFS in patients randomly assigned to undergo observation (77%; 90% CI, 71.9%–82.1%) versus completion lymphadenectomy (74.9%; 90% CI, 69.5%–80.3%) (HR, 1.03; 90% CI 0.71-1.50, P = 0.87).
  - At 3 years, the OS rates were similar between patients randomly assigned to undergo observation (81.7%; 90% CI, 76.8%–86.6%) versus completion lymphadenectomy (81.2%; 90% CI, 76.1%–86.3%) (HR, 0.96; 90% CI, 0.67–1.38; P = .87), although the trial was closed early due to low event rates.
  - In an exploratory analysis of DMFS in patients with micrometastasis thicker than 1 mm, there was no difference between the treatment groups (HR, 1.03; 90% CI, 0.63–1.71).

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Veronesi U, Cascinelli N: Narrow excision (1-cm margin). A safe procedure for thin cutaneous melanoma. Arch Surg 126 (4): 438-41, 1991.2009058 91181985
Veronesi U, Cascinelli N, Adamus J, et al.: Thin stage I primary cutaneous malignant melanoma. Comparison of excision with margins of 1 or 3 cm. N Engl J Med 318 (18): 1159-62, 1988.3079582 88202029
Cohn-Cedermark G, Rutqvist LE, Andersson R, et al.: Long term results of a randomized study by the Swedish Melanoma Study Group on 2-cm versus 5-cm resection margins for patients with cutaneous melanoma with a tumor thickness of 0.8-2.0 mm. Cancer 89 (7): 1495-501, 2000.11013363 20469241
Khayat D, Rixe O, Martin G, et al.: Surgical margins in cutaneous melanoma (2 cm versus 5 cm for lesions measuring less than 2.1-mm thick). Cancer 97 (8): 1941-6, 2003.12673721
Balch CM, Urist MM, Karakousis CP, et al.: Efficacy of 2-cm surgical margins for intermediate-thickness melanomas (1 to 4 mm). Results of a multi-institutional randomized surgical trial. Ann Surg 218 (3): 262-7; discussion 267-9, 1993.8373269 93384413
Haydu LE, Stollman JT, Scolyer RA, et al.: Minimum Safe Pathologic Excision Margins for Primary Cutaneous Melanomas (1-2 mm in Thickness): Analysis of 2131 Patients Treated at a Single Center. Ann Surg Oncol 23 (4): 1071-81, 2016.25956574
Hudson LE, Maithel SK, Carlson GW, et al.: 1 or 2 cm margins of excision for T2 melanomas: do they impact recurrence or survival? Ann Surg Oncol 20 (1): 346-51, 2013.23010731
Hochwald SN, Coit DG: Role of elective lymph node dissection in melanoma. Semin Surg Oncol 14 (4): 276-82, 1998.9588720 98248134
Essner R, Conforti A, Kelley MC, et al.: Efficacy of lymphatic mapping, sentinel lymphadenectomy, and selective complete lymph node dissection as a therapeutic procedure for early-stage melanoma. Ann Surg Oncol 6 (5): 442-9, 1999 Jul-Aug.10458681 99385863
Gershenwald JE, Thompson W, Mansfield PF, et al.: Multi-institutional melanoma lymphatic mapping experience: the prognostic value of sentinel lymph node status in 612 stage I or II melanoma patients. J Clin Oncol 17 (3): 976-83, 1999.10071292 99168850
Mraz-Gernhard S, Sagebiel RW, Kashani-Sabet M, et al.: Prediction of sentinel lymph node micrometastasis by histological features in primary cutaneous malignant melanoma. Arch Dermatol 134 (8): 983-7, 1998.9722728 98389952
Morton DL, Thompson JF, Cochran AJ, et al.: Sentinel-node biopsy or nodal observation in melanoma. N Engl J Med 355 (13): 1307-17, 2006.17005948
Faries MB, Thompson JF, Cochran AJ, et al.: Completion Dissection or Observation for Sentinel-Node Metastasis in Melanoma. N Engl J Med 376 (23): 2211-2222, 2017.28591523
Leiter U, Stadler R, Mauch C, et al.: Complete lymph node dissection versus no dissection in patients with sentinel lymph node biopsy positive melanoma (DeCOG-SLT): a multicentre, randomised, phase 3 trial. Lancet Oncol 17 (6): 757-767, 2016.27161539
Morton DL, Thompson JF, Cochran AJ, et al.: Final trial report of sentinel-node biopsy versus nodal observation in melanoma. N Engl J Med 370 (7): 599-609, 2014.24521106

## Treatment of Stage II Melanoma

### Treatment Options for Stage II Melanoma

Treatment options for stage II melanoma include:

1. Excision with lymph node management.
2. Adjuvant therapy.
  a. Immunotherapy.
    - Checkpoint inhibitors.
      - Pembrolizumab.

#### Excision

Evidence suggests that lesions no thicker than 2 mm (pT2b) may be treated conservatively with clinical radial excision margins of 1 cm to 2 cm. The decision to pursue a 1-cm versus 2-cm margin should be based on patient and lesion factors, including functional and cosmetic limitations. Evidence suggests that for melanomas measuring 2 mm or thicker (pT3a/b, pT4a/b), clinical radial margins of 2 cm are recommended. There is no evidence to support that a wider margin is beneficial.[1]

Evidence (excision):

1. The Intergroup Melanoma Surgical Trial Task 2b compared 2-cm versus 4-cm margins for 740 patients with melanomas that were 1 mm to 4 mm thick.[2]
  - With a median follow-up of more than 10 years, no significant difference in local recurrence or survival was observed between the two groups.
  - The reduction in margins from 4 cm to 2 cm was associated with a statistically significant reduction in the need for skin grafting (from 46% to 11%; P < .001).
2. A study conducted in the United Kingdom randomly assigned patients with melanomas thicker than 2 mm to undergo excision with either 1-cm or 3-cm margins.[3,4][Level of evidence A1]
  - At a median follow-up of 5 years, patients who underwent excision with 1-cm margins had higher rates of locoregional recurrence (hazard ratio [HR], 1.34; 95% confidence interval [CI], 1.06–1.71; P = .02).
  - No difference in overall survival (OS) was seen (HR, 0.81; 95% CI, 0.58–1.13; P = .386) between the two groups. However, at 8.8 years, there was a melanoma-specific survival advantage for patients who underwent excision with 3-cm margins compared with 1-cm margins (HR, 1.24; 95% CI, 1.01–1.52; P = .036).
  - This study suggests that 1-cm margins may not be adequate for patients with melanomas thicker than 2 mm.
3. In a multicenter international trial (NCT03638492 (https://www.cancer.gov/clinicaltrials/NCT03638492)), the Swedish and Danish melanoma groups randomly assigned patients with localized cutaneous melanoma thicker than 2mm to undergo excision with clinical margins of either 2 cm (n = 471) or 4 cm (n = 465).[1][Level of evidence A1]
  - With a median follow-up of 19.6 years, no significant difference in OS or melanoma-specific survival was observed between the two groups (HR, 0.98; 95% CI, 0.83–1.14; P = .75).

##### Lymph node management

###### Lymphatic mapping and sentinel lymph node biopsy (SLNB)

Lymphatic mapping and SLNB have assessed the presence of occult metastasis in the regional lymph nodes of patients with stage II disease. These procedures may identify individuals who can avoid regional lymph node dissection and individuals who may benefit from adjuvant therapy.[5-9]

To ensure accurate identification of the sentinel lymph node, lymphatic mapping and removal of the sentinel lymph node are performed during the same operation as the wide excision of the primary melanoma.

With the use of a vital blue dye and a radiopharmaceutical agent injected at the site of the primary tumor, the first lymph node in the lymphatic basin that drains the lesion can be identified, removed, and examined microscopically. Multiple studies have demonstrated the diagnostic accuracy of SLNB, with false-negative rates of 0% to 2%.[5,10-14]

###### Regional lymphadenectomy

In patients with microscopic melanoma in regional lymph nodes, immediate completion lymphadenectomy has widely been replaced by active observation, as long as close follow-up with nodal ultrasound surveillance can be achieved.[15,16] Completion lymphadenectomy may still be considered on a case-by-case basis.

Evidence (completion lymphadenectomy vs. observation with serial ultrasound of draining nodal basin):

1. The Multicenter Selective Lymphadenectomy Trial II (MSLT-II (https://www.cancer.gov/clinicaltrials/NCT00297895) [NCT00297895]) included 1,934 patients with primary melanomas and a positive sentinel node(s). Patients were randomly assigned to undergo either completion lymphadenectomy (n = 967) or nodal observation with ultrasound (n = 967). The primary end point was melanoma-specific survival.[15][Level of evidence A1]
  - After a follow-up of 3 years, there was no melanoma-specific survival advantage for patients randomly assigned to undergo completion lymphadenectomy versus nodal observation with ultrasound and delayed lymphadenectomy for subsequent nodal recurrence (86% [±1.3%] vs. 86% [±1.2%]; HR, 1.08; 95% CI, 0.88–1.34; P = .42).
  - At 3 years, the rate of nodal recurrence was 69% lower in the dissection group than in the observation group, with regional nodal disease control rates of 92% (±1.0%) versus 77% (±1.5%), respectively (HR, 0.31; 95% CI, 0.24–0.41; P < .001).
  - With a median follow-up of 43 months, there was no significant difference in distant metastasis–free survival (DMFS) between the two groups (HR, 1.10; 95% CI, 0.92–1.31; P = .31).
  - Adverse events were more common among the surgical cohort. Specifically, lymphedema occurred in 24.1% of patients in the dissection group versus 6.3% of patients in the observation group (P < .0001).
  - A subgroup analysis did not identify any group (i.e., patients with >1 positive sentinel lymph node or a sentinel lymph node tumor diameter >1 mm) that would benefit from a complete lymph node dissection.
2. The DeCOG-SLT (https://www.cancer.gov/clinicaltrials/NCT02434107) trial (NCT02434107) included 483 patients with primary melanoma and microscopically detected nodal metastases. Patients were randomly assigned to undergo completion lymphadenectomy (n = 240) or observation (n = 233). The primary end point was DMFS.[16][Level of evidence B1]
  - At a median follow-up of 35.5 months, there was no difference in DMFS between patients randomly assigned to undergo observation (77%; 90% CI, 71.9%–82.1%) versus completion lymphadenectomy (74.9%; 90% CI, 69.5%–80.3%) (HR, 1.03; 90% CI, 0.71–1.50; P = .87).
  - At 3 years, the OS rates were similar between patients randomly assigned to undergo observation (81.7%; 90% CI, 76.8%–86.6%) versus completion lymphadenectomy (81.2%; 90% CI, 76.1%–86.3%) (HR, 0.96; 90% CI, 0.67–1.38; P = .87), although the trial was closed early due to low event rates.
  - In an exploratory analysis of DMFS in patients with micrometastasis thicker than 1 mm, there was no difference between the treatment groups (HR, 1.03; 90% CI, 0.63–1.71).

#### Adjuvant therapy

Adjuvant therapeutic options are expanding for patients at high risk of recurrence after complete resection. Patients with resected stage IIB or stage IIC melanoma, despite not having lymph node involvement, have a similar risk of recurrence and melanoma-specific death as patients with stage III melanoma. As outlined in the Treatment of Resectable Stage III Melanoma section, the U.S. Food and Drug Administration (FDA) has approved several agents as adjuvant therapy for patients with resected stage III melanoma.

##### Immunotherapy

Adjuvant immunotherapy has demonstrated a recurrence-free survival (RFS) and DMFS benefit in patients with high-risk stage II melanoma that has been resected. These results led to FDA approval for the anti–programmed death-1 agent pembrolizumab. Data regarding potential OS benefit are still pending.

###### Checkpoint inhibitors

###### Pembrolizumab

Evidence (pembrolizumab):

1. In a multinational double-blind trial (KEYNOTE-716 (https://www.cancer.gov/clinicaltrials/NCT03553836) [NCT03553836]), patients with completely resected stage IIB or stage IIC melanoma were randomly assigned (1:1) to receive either pembrolizumab or placebo. The primary end point was RFS, defined as the time from randomization until the date of first recurrence or death from any cause. If recurrence was documented, patients could cross over or repeat treatment with pembrolizumab. The secondary end point was DMFS. Pembrolizumab was given as an intravenous infusion of 200 mg every 3 weeks, for a total of 17 doses (approximately 1 year).
  A total of 976 patients were randomly assigned: 487 to pembrolizumab and 489 to placebo. Baseline characteristics were balanced, including the number of patients with ulcerated tumors (40% of stage IIB; 36% of stage IIC) in both arms.[17]
  - At the first interim analysis with a median follow-up of 14.4 months, the 12-month RFS rate was 90.0% (95% CI, 87%–93%) in the pembrolizumab group and 83% (95% CI, 79%–86%) in the placebo group.[17][Level of evidence B1]
  - At the second interim analysis with a median follow-up of 20.9 months, the 18-month RFS rate was 86% (95% CI, 82%–89%) in the pembrolizumab group and 77% (95% CI, 73%–81%) in the placebo group.
  - At a median follow-up of 39.4 months, the 36-month RFS rate was 76.2% in the pembrolizumab group and 63.4% in the placebo group. An updated analysis of DMFS reported a 36-month DMFS rate of 84.4% in the pembrolizumab group and 74.7% in the placebo group. Median DMFS was not reached in either group.[18,19]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Utjés D, Malmstedt J, Teras J, et al.: 2-cm versus 4-cm surgical excision margins for primary cutaneous melanoma thicker than 2 mm: long-term follow-up of a multicentre, randomised trial. Lancet 394 (10197): 471-477, 2019.31280965
Balch CM, Urist MM, Karakousis CP, et al.: Efficacy of 2-cm surgical margins for intermediate-thickness melanomas (1 to 4 mm). Results of a multi-institutional randomized surgical trial. Ann Surg 218 (3): 262-7; discussion 267-9, 1993.8373269 93384413
Thomas JM, Newton-Bishop J, A'Hern R, et al.: Excision margins in high-risk malignant melanoma. N Engl J Med 350 (8): 757-66, 2004.14973217
Hayes AJ, Maynard L, Coombes G, et al.: Wide versus narrow excision margins for high-risk, primary cutaneous melanomas: long-term follow-up of survival in a randomised trial. Lancet Oncol 17 (2): 184-192, 2016.26790922
Gershenwald JE, Thompson W, Mansfield PF, et al.: Multi-institutional melanoma lymphatic mapping experience: the prognostic value of sentinel lymph node status in 612 stage I or II melanoma patients. J Clin Oncol 17 (3): 976-83, 1999.10071292 99168850
McMasters KM, Reintgen DS, Ross MI, et al.: Sentinel lymph node biopsy for melanoma: controversy despite widespread agreement. J Clin Oncol 19 (11): 2851-5, 2001.11387357 21281035
Cherpelis BS, Haddad F, Messina J, et al.: Sentinel lymph node micrometastasis and other histologic factors that predict outcome in patients with thicker melanomas. J Am Acad Dermatol 44 (5): 762-6, 2001.11312421 21211465
Essner R: The role of lymphoscintigraphy and sentinel node mapping in assessing patient risk in melanoma. Semin Oncol 24 (1 Suppl 4): S8-10, 1997.9122735 97252930
Chan AD, Morton DL: Sentinel node detection in malignant melanoma. Recent Results Cancer Res 157: 161-77, 2000.10857170 20315159
Morton DL, Wen DR, Wong JH, et al.: Technical details of intraoperative lymphatic mapping for early stage melanoma. Arch Surg 127 (4): 392-9, 1992.1558490 92215101
Reintgen D, Cruse CW, Wells K, et al.: The orderly progression of melanoma nodal metastases. Ann Surg 220 (6): 759-67, 1994.7986143 95077477
Thompson JF, McCarthy WH, Bosch CM, et al.: Sentinel lymph node status as an indicator of the presence of metastatic melanoma in regional lymph nodes. Melanoma Res 5 (4): 255-60, 1995.7496161 96120291
Uren RF, Howman-Giles R, Thompson JF, et al.: Lymphoscintigraphy to identify sentinel lymph nodes in patients with melanoma. Melanoma Res 4 (6): 395-9, 1994.7703720 95218465
Bostick P, Essner R, Glass E, et al.: Comparison of blue dye and probe-assisted intraoperative lymphatic mapping in melanoma to identify sentinel nodes in 100 lymphatic basins. Arch Surg 134 (1): 43-9, 1999.9927129 99124319
Faries MB, Thompson JF, Cochran AJ, et al.: Completion Dissection or Observation for Sentinel-Node Metastasis in Melanoma. N Engl J Med 376 (23): 2211-2222, 2017.28591523
Leiter U, Stadler R, Mauch C, et al.: Complete lymph node dissection versus no dissection in patients with sentinel lymph node biopsy positive melanoma (DeCOG-SLT): a multicentre, randomised, phase 3 trial. Lancet Oncol 17 (6): 757-767, 2016.27161539
Luke JJ, Rutkowski P, Queirolo P, et al.: Pembrolizumab versus placebo as adjuvant therapy in completely resected stage IIB or IIC melanoma (KEYNOTE-716): a randomised, double-blind, phase 3 trial. Lancet 399 (10336): 1718-1729, 2022.35367007
Long GV, Luke JJ, Khattak MA, et al.: Pembrolizumab versus placebo as adjuvant therapy in resected stage IIB or IIC melanoma (KEYNOTE-716): distant metastasis-free survival results of a multicentre, double-blind, randomised, phase 3 trial. Lancet Oncol 23 (11): 1378-1388, 2022.36265502
Luke JJ, Ascierto PA, Khattak MA, et al.: Pembrolizumab Versus Placebo as Adjuvant Therapy in Resected Stage IIB or IIC Melanoma: Final Analysis of Distant Metastasis-Free Survival in the Phase III KEYNOTE-716 Study. J Clin Oncol 42 (14): 1619-1624, 2024.38452313

## Treatment of Resectable Stage III Melanoma

### Treatment Options for Resectable Stage III Melanoma

Treatment options for resectable stage III melanoma include the following:

1. Excision with or without lymph node management.
2. Neoadjuvant therapy.
  a. Immunotherapy.
    - Checkpoint inhibitors.
      - Pembrolizumab.
      - Ipilimumab and nivolumab.
3. Adjuvant therapy.
  a. Immunotherapy.
    - Checkpoint inhibitors.
      - Nivolumab.
      - Pembrolizumab.
      - Ipilimumab.
  b. Combination signal transduction inhibitors.
    - Dabrafenib plus trametinib.
4. Combination immunotherapies, including vaccines (under clinical evaluation).
5. Adjuvant therapies that target a known pathogenic variant (e.g., KIT) (under clinical evaluation).
6. Intralesional therapies (under clinical evaluation).

#### Excision

The primary tumor may be treated with wide local excision with 1-cm to 2-cm margins, depending on tumor thickness and location.[1-7] Skin grafting may be necessary to close the resulting defect.

##### Lymph node management

###### Sentinel lymph node biopsy (SLNB)

Lymphatic mapping and SLNB can be considered to assess the presence of occult metastases in the regional lymph nodes of patients with primary tumors measuring at least 0.8 mm thick. These procedures may identify individuals who can avoid regional lymph node dissection and individuals who may benefit from adjuvant therapy.[3,8-12]

To ensure accurate identification of the sentinel lymph node, lymphatic mapping and removal of the sentinel lymph node are performed during the same operation as the wide excision of the primary melanoma.

Multiple studies have demonstrated the diagnostic accuracy of SLNB, with false-negative rates of 0% to 2%.[8,12-17] If micrometastatic melanoma is detected, active surveillance with ultrasound of the draining nodal basin is an acceptable treatment recommendation that has widely replaced complete lymph node dissection (CLND).[18,19] A complete regional lymphadenectomy can be considered in select populations.

###### Regional lymphadenectomy

In patients with microscopic melanoma in regional lymph nodes, immediate completion lymphadenectomy has widely been replaced by active observation, as long as close follow-up with nodal ultrasound surveillance can be achieved. Completion lymphadenectomy may still be considered on a case-by-case basis.

For patients who present with clinically detected (i.e., macroscopic) regional lymph node involvement in the absence of distant disease, therapeutic regional lymphadenectomy may be performed.

#### Neoadjuvant therapy

Resection of the bulk of the tumor and tumor-infiltrating lymphocytes may decrease the potential effect of programmed death-1 (PD-1) blockade in the adjuvant setting, leading investigators to study the use of neoadjuvant immunotherapy. Neoadjuvant pembrolizumab can be considered for patients with high-risk, node-positive disease or resectable metastatic disease. This treatment approach is based on the results of a randomized phase II trial in which 1 year of neoadjuvant and adjuvant pembrolizumab resulted in an improvement in event-free survival (EFS) compared with primary resection plus adjuvant pembrolizumab. The U.S. Food and Drug Administration (FDA) has not approved this regimen, pending the completion of a randomized phase III trial.

##### Immunotherapy

###### Checkpoint inhibitors

###### Pembrolizumab

Evidence (pembrolizumab):

1. An open-label phase II study (SWOG S1801 (https://www.cancer.gov/clinicaltrials/NCT03698019) [NCT03698019]) conducted at 90 sites in the United States enrolled 313 patients with resectable macroscopic stage IIIB to stage IV melanoma. Patients were randomly assigned (1:1) to receive either three cycles of neoadjuvant pembrolizumab (200 mg intravenously [IV] every 3 weeks) followed by surgery and fifteen cycles of adjuvant pembrolizumab (n = 154 patients) or primary surgery followed by eighteen cycles of adjuvant pembrolizumab (n = 159 patients).[20] The primary end point was EFS in the intention-to-treat population. Events were defined as disease progression or toxic effects that precluded surgery; the inability to resect all gross disease; disease progression, surgical complications, or toxic effects of treatment that precluded the initiation of adjuvant therapy within 84 days after surgery; recurrence of melanoma after surgery; or death from any cause. Exclusion criteria included prior immunotherapy for melanoma, active autoimmune disease in patients who had received systemic treatment within 2 years before trial entry, uveal melanoma, and any history of brain metastasis.
  - The median duration of follow-up was 14.7 months in both groups. A total of 105 events occurred (38 in the neoadjuvant-adjuvant group and 67 in the adjuvant-only group). EFS was significantly longer in the neoadjuvant-adjuvant group than in the adjuvant-only group (P = .004). The EFS rate at 2 years was 72% (95% confidence interval [CI], 64%–80%) in the neoadjuvant-adjuvant group and 49% (95% CI, 41%–59%) in the adjuvant-only group.[20][Level of evidence B1]
  - At the time of data cutoff, 36 deaths (14 in the neoadjuvant-adjuvant group and 22 in the adjuvant-only group) were reported. This small number of deaths precluded a comparison of overall survival (OS). The benefit of neoadjuvant-adjuvant pembrolizumab was seen across all subgroups of patients including those with BRAF pathogenic variants.
  - Among the 152 patients in the neoadjuvant–adjuvant group who had received at least one dose of pembrolizumab, 11 (7%) had at least one grade 3 or 4 adverse event that was deemed by the investigators to be related to pembrolizumab. The incidence of adverse events of grade 3 or higher during adjuvant therapy was similar in the two groups (12% in the neoadjuvant-adjuvant group and 14% in the adjuvant-only group). No new toxic effects of pembrolizumab were observed in either trial group. No deaths attributed by the investigators to pembrolizumab occurred in either group.

###### Ipilimumab and nivolumab

Evidence (ipilimumab and nivolumab):

1. An open-label phase III study (NADINA (https://www.cancer.gov/clinicaltrials/NCT04949113) [NCT04949113]) included patients with resectable macroscopic stage III melanoma. Patients were randomly assigned (1:1) to receive either two cycles of neoadjuvant ipilimumab plus nivolumab every 3 weeks, followed by lymph node dissection/resection of in-transit metastases or lymph node dissection followed by 12 cycles of adjuvant nivolumab every 4 weeks. A total of 423 eligible patients were randomly assigned (212 patients to the neoadjuvant group and 211 to the adjuvant-only group). Adjuvant therapy for patients assigned to the neoadjuvant group was dictated by pathological response. Patients who had a major pathological response (≤10% residual viable tumor) did not receive any adjuvant treatment. Patients who had a pathological partial response (11%–50%) or a pathological nonresponse (>50% residual tumor) received either adjuvant dabrafenib plus trametinib for 46 weeks or an additional 11 cycles of adjuvant nivolumab. The primary end point was EFS in the intention-to-treat population. Events were defined as the time from randomization to the occurrence of progression to unresectable melanoma before surgery, disease recurrence, or death due to melanoma or treatment.[21]
  - The median duration of follow-up was 10.6 months in both groups. A total of 100 events occurred (28 in the neoadjuvant-adjuvant group and 72 in the adjuvant-only group). EFS was significantly longer in the neoadjuvant group than in the adjuvant-only group. The 12-month EFS rate was 83.7% (95% CI, 73.8%–94.8%) in the neoadjuvant group and 57.2% (95% CI, 45.1%–72.7%) in the adjuvant-alone group.[21][Level of evidence B1] The benefit of neoadjuvant therapy was seen across all subgroups of patients, including those with BRAF pathogenic variants.
  - Among the 212 patients in the neoadjuvant group who received at least one dose of treatment, 47.2% had at least one grade 3 or 4 adverse event, compared with 34.1% in the adjuvant-only group. No new toxic effects of ipilimumab and nivolumab were observed in either trial group. One patient in the adjuvant group died of pneumonitis caused by treatment. No treatment-related deaths occurred in the neoadjuvant group.

#### Adjuvant therapy

Adjuvant therapeutic options are expanding for patients at high risk of recurrence after complete resection and include checkpoint inhibitors and combination signal transduction inhibitor therapy. Ipilimumab was the first checkpoint inhibitor to be approved by the FDA as adjuvant therapy. It has demonstrated improved OS when given at 10 mg/kg (ipi10), compared with placebo (EORTC 18071 (https://www.cancer.gov/clinicaltrials/NCT00636168) [NCT00636168]).[22] However, ipi10 has significant toxicity at this dose. The North American Intergroup Trial E1609 (https://www.cancer.gov/clinicaltrials/NCT01274338) (NCT01274338), designed with three treatment groups, compared ipi10 with ipilimumab at a lower dose of 3 mg/kg (ipi3) (approved for metastatic disease) and with high-dose interferon (HDI). Patients who received ipi3 had a significant improvement in OS compared with ipi10.[23] These data do not support HDI as an adjuvant treatment option for melanoma. As newer checkpoint inhibitors emerge, the role of ipi3 remains to be further defined.

Large randomized trials with the newer checkpoint inhibitors (nivolumab and pembrolizumab) and with combination signal transduction inhibitors (dabrafenib plus trametinib) showed a clinically significant impact on relapse-free survival (RFS). The CheckMate 238 (https://www.cancer.gov/clinicaltrials/NCT02388906) (NCT02388906) trial compared nivolumab with ipi10 and found that nivolumab produced superior RFS and had a more tolerable safety profile.[24] Pembrolizumab produced superior RFS compared with placebo, with data on OS still maturing in the MK-3475-054/KEYNOTE-054 (https://www.cancer.gov/clinicaltrials/NCT02362594) trial (NCT02362594).[25] Dabrafenib plus trametinib produced superior RFS compared with placebo, with data on OS still maturing in the COMBI-AD (https://www.cancer.gov/clinicaltrials/NCT01682083) trial (NCT01682083).[26] Single-agent BRAF-inhibitor therapy with vemurafenib did not show improved RFS compared with placebo in the BRIM8 (https://www.cancer.gov/clinicaltrials/NCT01667419) trial (NCT01667419).[27]

The benefit of immunotherapy with ipilimumab, nivolumab, and pembrolizumab has been seen regardless of programmed death-ligand 1 (PD-L1) expression or the presence of BRAF pathogenic variants. Combination signal transduction inhibitor therapy with dabrafenib plus trametinib is an additional option for patients with BRAF variants.

Patients should consider participating in clinical trials to identify treatments that will further extend RFS and OS with less toxicity and shorter treatment schedules.

##### Immunotherapy

###### Checkpoint inhibitors

###### Nivolumab

Evidence (nivolumab):

1. In a multinational double-blind trial (CheckMate 238 (https://www.cancer.gov/clinicaltrials/NCT02388906) [NCT02388906]), patients with stage IIIB, IIIC, or IV melanoma who underwent complete resection were randomly assigned (1:1) to receive either nivolumab or ipilimumab.[24][Level of evidence B1] The primary end point was RFS and was defined as time from randomization until the date of the first recurrence, new primary melanoma, or death from any cause. Patients who were excluded included those with resection occurring more than 12 weeks before randomization, autoimmune disease, use of systemic glucocorticoids, previous systemic therapy for melanoma, and an Eastern Cooperative Oncology Group (ECOG) Performance Status (PS) score higher than 1. Nivolumab (3 mg/kg) was given IV every 2 weeks and ipilimumab (10 mg/kg) was given every 3 weeks for four doses, then every 3 months for up to 1 year or until disease recurrence, along with corresponding placebo.
  A total of 906 patients were randomly assigned: 453 patients to nivolumab and 453 patients to ipilimumab. Baseline characteristics were balanced in the two treatment groups. Approximately 81% of patients had stage III disease, 32% had ulcerated primary melanoma, 48% had macroscopic lymph node involvement, 62% had less than a 5% PD-L1 expression, and 42% had BRAF pathogenic variants.
  - The European Organisation for Research and Treatment of Cancer (EORTC) Independent Data Monitoring Committee stopped the study at the protocol-specified interim analysis, when all patients had a minimum follow-up of 18 months, at which time there were 360 events of RFS. The median RFS has not been reached in either treatment group. At 12 months, the RFS rate was 70.5% (95% CI, 66.1%–74.0%) for patients treated with nivolumab versus 60.8% (95% CI, 56.0%–65.2%) for patients treated with ipilimumab. Recurrence or death occurred in 34% (154 of 453) of patients treated with nivolumab versus 45.5% (206 of 453) of patients treated with ipilimumab (hazard ratio [HR] _recurrence or death_, 0.65; 97.56% CI, 0.51–0.83; P < .001). Subgroup analyses of RFS favored nivolumab regardless of PD-L1 expression or the presence of a BRAF V600 pathogenic variant.
  - Patients treated with nivolumab had fewer adverse events, including grade 3 to 4 serious adverse events and death. Adverse events led to treatment discontinuation in 9.7% of patients assigned to nivolumab and 42.6% of patients assigned to ipilimumab. Two treatment-related deaths occurred among patients treated with ipilimumab (e.g., marrow aplasia and colitis) and none occurred among the patients treated with nivolumab. The adverse event profile was like the type of checkpoint inhibitor toxicities seen in the metastatic setting, with immune-related events most commonly seen in the gastrointestinal system, hepatic system, and skin. Grade 3 or 4 adverse events occurred in 14% of patients treated with nivolumab and in 46% of patients treated with ipilimumab.
  - An updated analysis, after a minimum of 4 years of follow-up, showed an RFS rate of 51.7% (95% CI, 46.8%–56.3%) for patients who received nivolumab versus 41.2% (95% CI, 36.4%–45.9%) for patients who received ipilimumab (HR _relapse or death_, 0.71; 95% CI, 0.60–0.86; P = .0003). Median OS has not been reached in either group.[28]

###### Pembrolizumab

Evidence (pembrolizumab):

1. In a multinational double-blind trial (MK-3475-054/KEYNOTE-054 (https://www.cancer.gov/clinicaltrials/NCT02362594) [NCT02362594]), patients with completely resected stage IIIA, IIIB, or IIIC melanoma were randomly assigned (1:1) to receive either pembrolizumab or placebo.[25][Level of evidence B1] The primary end point was RFS, defined as time from randomization until the date of first recurrence or death from any cause. If recurrence was documented, patients could cross over or repeat treatment with pembrolizumab. Pembrolizumab was given as an IV infusion of 200 mg every 3 weeks, for a total of 18 doses (approximately 1 year).
  A total of 1,019 patients were randomly assigned: 514 to pembrolizumab and 505 to placebo. Baseline characteristics were balanced in the two treatment groups. Approximately 40% had ulcerated primary melanoma, 66% had macroscopic lymph node involvement, 84% had positive PD-L1 expression (melanoma score >2 by 22C3 antibody assay), and 44% had BRAF pathogenic variants.
  - The EORTC Independent Data Monitoring Committee reviewed the unblinded results at an amended interim analysis when 351 events (recurrences or deaths) had occurred. The results were positive, and the interim analysis of RFS became the final analysis.
  - At the amended interim analysis with a median follow-up of 15 months, the 12-month RFS rate was 75.4% (95% CI, 71.3%–78.9%) in the pembrolizumab group versus 61.0% (95% CI, 56.5%–65.1%) in the placebo group.
  - An update of the primary end point of RFS with a median follow-up 3.5 years showed an RFS rate of 59.8% (95% CI, 55.3%–64.1%) in the pembrolizumab group versus 41.4% (95% CI, 39.2%–48.8%) in the placebo group (HR, 0.59; 95% CI, 0.49–0.73).[29]
  - Pembrolizumab maintained its effect regardless of PD-L1 expression or BRAF pathogenic variant status.
  - Approximately 14% of patients discontinued pembrolizumab due to an adverse event. Grade 3, 4, or 5 adverse events considered to be related to pembrolizumab occurred in 15% of patients. There was one death due to treatment (myositis).

###### Ipilimumab

Evidence (ipilimumab):

1. The open-label, three-arm, North American Intergroup trial E1609 (https://www.cancer.gov/clinicaltrials/NCT01274338) (NCT01274338) compared two doses of ipilimumab with HDI as adjuvant therapy in high-risk patients with melanoma.[23] A total of 1,670 patients with resected disease (defined by the American Joint Committee on Cancer, 7th edition, as stage IIIB, IIIC, M1a, or M1b) were randomly assigned (1:1:1) to ipi3 or ipi10 every 3 weeks for four doses (induction), followed by the same dose every 12 weeks for four doses (maintenance), or HDI 20 million units/m^2^ per day, 5 days per week for 4 weeks (induction), followed by 10 million units/m^2^ daily subcutaneously every other day, 3 days per week for 48 weeks (maintenance).[23][Level of evidence A1]
  The trial was designed with two coprimary end points, RFS and OS, with a hierarchic analysis to evaluate ipi3 versus HDI followed by ipi10 versus HDI. The time to event was longer than anticipated and the design was amended for a final analysis at a data cutoff date giving a median follow-up time of 57.4 months (range, 0.03−86.6).
  - Ipi3 significantly improved OS compared with HDI (HR, 0.78; 95% repeated CI, 0.61−0.99; P = .044), but not RFS (HR, 0.85; 95% CI, 0.66−1.09; P = .065).
  - Ipi10 did not significantly improve OS or RFS compared with HDI (HR, 0.88; 95.6% CI, 0.69−1.12 and exploratory HR, 0.84; 99.4% CI, 0.65−1.09, respectively).
  - Salvage treatments were used in 69.7% of patients after ipi3, 51.6% of patients after ipi10, and 86.2% of patients after HDI.
  Toxicity with ipi3 was lower than with ipi10; however, both had treatment-related discontinuations and death.
  - Treatment-related discontinuations occurred in 34.9% of the ipi3 group and in 54.1% of the ipi10 group.
  - Three possibly treatment-related deaths occurred in the ipi3 group, five in the ipi10 group, and two in the HDI group.
  The study concluded that evidence no longer supports a role for HDI as adjuvant therapy for patients with high-risk melanoma. Further, ipi3 provides OS data superior to ipi10 compared with HDI. The role of ipilimumab as adjuvant monotherapy is unclear because the CheckMate 238 trial demonstrated that nivolumab was superior to ipi10 in improving RFS, with OS data still maturing.
2. In a multinational double-blind trial (EORTC 18071 [NCT00636168]), patients with stage III melanoma, who had complete resection, were randomly assigned (1:1) to receive either ipilimumab or placebo.[30][Level of evidence B1] Exclusion criteria comprised patients with lymph node metastasis larger than 1 mm, in-transit metastasis, resection occurring more than 12 weeks before randomization, autoimmune disease, previous or concurrent immunosuppressive therapy, previous systemic therapy for melanoma, and an ECOG PS score higher than 1. The ipilimumab dose was 10 mg/kg every 3 weeks for four doses, then every 3 months for up to 3 years. The primary end point was RFS, defined as recurrence or death (regardless of cause), whichever came first, as assessed by an independent review committee.
  - A total of 951 patients were enrolled (475 patients to the ipilimumab arm and 476 patients to the placebo arm). The median age was 51 years, and 94% of the patients had a PS of 0.
  - At a median follow-up of 2.7 years, there were 528 RFS events: 234 in the ipilimumab group (49%; 220 recurrences, 14 deaths) and 294 in the placebo group (62%; 289 recurrences, 5 deaths). Median RFS was 26 months for the ipilimumab group (95% CI, 19–39) versus 17 months for the placebo group (95% CI, 13–22). The HR was 0.75 (95% CI, 0.64–0.90; P < .002). The effect of ipilimumab was consistent across subgroups.
  - Ipilimumab was discontinued because of adverse events in 52% of the patients. Patients received ipilimumab for a median of four doses; 36% of patients in the ipilimumab group stayed on treatment for more than 6 months, and 26% stayed on treatment for more than 1 year. Five patients died from drug-related events: three secondary to colitis, one with myocarditis, and one of multiorgan failure with Guillain-Barré syndrome. The most common adverse events were gastrointestinal, hepatic, and endocrine related and included rash, fatigue, and headache.
  An updated analysis was performed at a median follow-up of 5.3 years.[22]
  - The 5-year RFS rate was 40.8% in patients treated with ipilimumab and 30.3% in patients who received the placebo (HR _recurrence or death_, 0.76; 95% CI, 0.64–0.89; P < .001). The median RFS rate was 27.6% in patients treated with ipilimumab and 17.1% in patients who received the placebo.
  - The 5-year OS rate, a secondary end point, was 65.4% in patients treated with ipilimumab versus 54.4% in patients who received the placebo (HR_death_, 0.72; 95.1% CI, 0.58–0.88; P = .001).

Data from this trial (EORTC 18071), which tested high-dose ipilimumab at 10 mg/kg compared with placebo, served as the basis for the approval of ipilimumab in the adjuvant setting. However, the subsequent intergroup trial, E1609 (described above), demonstrated better outcomes with low-dose (3 mg/kg) ipilimumab, which is also the dose approved for metastatic disease.

##### Combination signal transduction inhibitors

###### Dabrafenib plus trametinib

Evidence (dabrafenib plus trametinib):

1. A multinational double-blind trial (COMBI-AD (https://www.cancer.gov/clinicaltrials/NCT01682083) [NCT01682083]) included patients with stage IIIA, IIIB, or IIIC melanoma with BRAF V600E or V600K pathogenic variants who underwent completion lymphadenectomy. Patients were randomly assigned (1:1) to receive either dabrafenib plus trametinib or two matched placebo tablets.[26] The primary end point was RFS, defined as time from randomization until the date of first recurrence or death from any cause. Patients with resection occurring more than 12 weeks before random assignment and an ECOG PS score higher than 1 were excluded. Dabrafenib was given at a dose of 150 mg twice daily plus trametinib at a dose of 2 mg once daily (combination therapy) for 12 months in the absence of disease recurrence, unacceptable toxic effects, or death. A total of 870 patients were randomly assigned (438 patients to combination therapy and 432 patients to placebo). Baseline characteristics were balanced in the two treatment groups. Most patients (91%) had BRAF V600E pathogenic variants compared with 9% who had BRAF V600K variants. Most patients (92%) had an ECOG PS of 0.
  - At the data cutoff date for the primary analysis, the minimum follow-up was 2.5 years (median, 2.8 years), and all patients had completed trial treatment. Disease recurrence occurred in 163 of 438 patients (37%) who received combination therapy and in 247 of 432 patients (57%) who received placebo (HR_relapse or death_, 0.47; 95% CI, 0.39–0.58; P < .001). Median RFS had not been reached in the combination arm (95% CI, 44.5–not reached) and was 16.6 months (95% CI, 12.7–22.1) in the placebo group.[26][Level of evidence B1]
  - In the combination therapy arm, 26% of the patients had an adverse event leading to the discontinuation of therapy, 38% required dose reduction, and 66% required dose interruption. In the placebo arm, 3% of the patients had an adverse event leading to discontinuation of therapy, 3% required dose reduction, and 15% required dose interruption. Serious adverse events occurred in 36% of the patients who received the combination therapy and 10% of the patients in the placebo group. One death, which resulted from pneumonia, was reported in the combination therapy arm.
  - A final analysis performed after a minimum of 8.33 years of follow-up showed superior RFS for patients who received the dabrafenib plus trametinib combination compared with patients who received placebo. Of patients who received the combination, 52% (95% CI, 47.4%–56.3%) were alive without relapse compared with 36% (95% CI, 30.9%–40.2%) of patients who received the placebo (HR, 0.52; 95% CI, 0.43–0.63). DMFS was also improved in patients who received the combination (60% vs. 46%; HR, 0.56; 95% CI, 0.44–0.71). An OS analysis showed improvement that was not statistically significant (HR, 0.80; 95% CI, 0.62–1.01).[31,32]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Veronesi U, Cascinelli N: Narrow excision (1-cm margin). A safe procedure for thin cutaneous melanoma. Arch Surg 126 (4): 438-41, 1991.2009058 91181985
Veronesi U, Cascinelli N, Adamus J, et al.: Thin stage I primary cutaneous malignant melanoma. Comparison of excision with margins of 1 or 3 cm. N Engl J Med 318 (18): 1159-62, 1988.3079582 88202029
Wagner JD, Gordon MS, Chuang TY, et al.: Current therapy of cutaneous melanoma. Plast Reconstr Surg 105 (5): 1774-99; quiz 1800-1, 2000.10809113 20267110
Cohn-Cedermark G, Rutqvist LE, Andersson R, et al.: Long term results of a randomized study by the Swedish Melanoma Study Group on 2-cm versus 5-cm resection margins for patients with cutaneous melanoma with a tumor thickness of 0.8-2.0 mm. Cancer 89 (7): 1495-501, 2000.11013363 20469241
Balch CM, Soong SJ, Smith T, et al.: Long-term results of a prospective surgical trial comparing 2 cm vs. 4 cm excision margins for 740 patients with 1-4 mm melanomas. Ann Surg Oncol 8 (2): 101-8, 2001.11258773 21156211
Heaton KM, Sussman JJ, Gershenwald JE, et al.: Surgical margins and prognostic factors in patients with thick (>4mm) primary melanoma. Ann Surg Oncol 5 (4): 322-8, 1998.9641453 98303155
Balch CM, Urist MM, Karakousis CP, et al.: Efficacy of 2-cm surgical margins for intermediate-thickness melanomas (1 to 4 mm). Results of a multi-institutional randomized surgical trial. Ann Surg 218 (3): 262-7; discussion 267-9, 1993.8373269 93384413
Shen P, Wanek LA, Morton DL: Is adjuvant radiotherapy necessary after positive lymph node dissection in head and neck melanomas? Ann Surg Oncol 7 (8): 554-9; discussion 560-1, 2000.11005552 20458562
Hochwald SN, Coit DG: Role of elective lymph node dissection in melanoma. Semin Surg Oncol 14 (4): 276-82, 1998.9588720 98248134
Cascinelli N, Morabito A, Santinami M, et al.: Immediate or delayed dissection of regional nodes in patients with melanoma of the trunk: a randomised trial. WHO Melanoma Programme. Lancet 351 (9105): 793-6, 1998.9519951 98178773
Koops HS, Vaglini M, Suciu S, et al.: Prophylactic isolated limb perfusion for localized, high-risk limb melanoma: results of a multicenter randomized phase III trial. European Organization for Research and Treatment of Cancer Malignant Melanoma Cooperative Group Protocol 18832, the World Health Organization Melanoma Program Trial 15, and the North American Perfusion Group Southwest Oncology Group-8593. J Clin Oncol 16 (9): 2906-12, 1998.9738557 98408937
Wong SL, Balch CM, Hurley P, et al.: Sentinel lymph node biopsy for melanoma: American Society of Clinical Oncology and Society of Surgical Oncology joint clinical practice guideline. J Clin Oncol 30 (23): 2912-8, 2012.22778321
Kirkwood JM, Strawderman MH, Ernstoff MS, et al.: Interferon alfa-2b adjuvant therapy of high-risk resected cutaneous melanoma: the Eastern Cooperative Oncology Group Trial EST 1684. J Clin Oncol 14 (1): 7-17, 1996.8558223 96140275
Kirkwood JM, Ibrahim JG, Sondak VK, et al.: High- and low-dose interferon alfa-2b in high-risk melanoma: first analysis of intergroup trial E1690/S9111/C9190. J Clin Oncol 18 (12): 2444-58, 2000.10856105 20314663
Eggermont AM, Suciu S, Santinami M, et al.: Adjuvant therapy with pegylated interferon alfa-2b versus observation alone in resected stage III melanoma: final results of EORTC 18991, a randomised phase III trial. Lancet 372 (9633): 117-26, 2008.18620949
Hancock BW, Wheatley K, Harris S, et al.: Adjuvant interferon in high-risk melanoma: the AIM HIGH Study--United Kingdom Coordinating Committee on Cancer Research randomized study of adjuvant low-dose extended-duration interferon Alfa-2a in high-risk resected malignant melanoma. J Clin Oncol 22 (1): 53-61, 2004.14665609
Chapman PB, Hauschild A, Robert C, et al.: Improved survival with vemurafenib in melanoma with BRAF V600E mutation. N Engl J Med 364 (26): 2507-16, 2011.21639808
Faries MB, Thompson JF, Cochran AJ, et al.: Completion Dissection or Observation for Sentinel-Node Metastasis in Melanoma. N Engl J Med 376 (23): 2211-2222, 2017.28591523
Leiter U, Stadler R, Mauch C, et al.: Complete lymph node dissection versus no dissection in patients with sentinel lymph node biopsy positive melanoma (DeCOG-SLT): a multicentre, randomised, phase 3 trial. Lancet Oncol 17 (6): 757-767, 2016.27161539
Patel SP, Othus M, Chen Y, et al.: Neoadjuvant-Adjuvant or Adjuvant-Only Pembrolizumab in Advanced Melanoma. N Engl J Med 388 (9): 813-823, 2023.36856617
Blank CU, Lucas MW, Scolyer RA, et al.: Neoadjuvant Nivolumab and Ipilimumab in Resectable Stage III Melanoma. N Engl J Med 391 (18): 1696-1708, 2024.38828984
Eggermont AM, Chiarion-Sileni V, Grob JJ, et al.: Prolonged Survival in Stage III Melanoma with Ipilimumab Adjuvant Therapy. N Engl J Med 375 (19): 1845-1855, 2016.27717298
Tarhini AA, Lee SJ, Hodi FS, et al.: Phase III Study of Adjuvant Ipilimumab (3 or 10 mg/kg) Versus High-Dose Interferon Alfa-2b for Resected High-Risk Melanoma: North American Intergroup E1609. J Clin Oncol 38 (6): 567-575, 2020.31880964
Weber J, Mandala M, Del Vecchio M, et al.: Adjuvant Nivolumab versus Ipilimumab in Resected Stage III or IV Melanoma. N Engl J Med 377 (19): 1824-1835, 2017.28891423
Eggermont AMM, Blank CU, Mandala M, et al.: Adjuvant Pembrolizumab versus Placebo in Resected Stage III Melanoma. N Engl J Med 378 (19): 1789-1801, 2018.29658430
Long GV, Hauschild A, Santinami M, et al.: Adjuvant Dabrafenib plus Trametinib in Stage III BRAF-Mutated Melanoma. N Engl J Med 377 (19): 1813-1823, 2017.28891408
Maio M, Lewis K, Demidov L, et al.: Adjuvant vemurafenib in resected, BRAFV600 mutation-positive melanoma (BRIM8): a randomised, double-blind, placebo-controlled, multicentre, phase 3 trial. Lancet Oncol 19 (4): 510-520, 2018.29477665
Ascierto PA, Del Vecchio M, Mandalá M, et al.: Adjuvant nivolumab versus ipilimumab in resected stage IIIB-C and stage IV melanoma (CheckMate 238): 4-year results from a multicentre, double-blind, randomised, controlled, phase 3 trial. Lancet Oncol 21 (11): 1465-1477, 2020.32961119
Eggermont AMM, Blank CU, Mandalà M, et al.: Adjuvant pembrolizumab versus placebo in resected stage III melanoma (EORTC 1325-MG/KEYNOTE-054): distant metastasis-free survival results from a double-blind, randomised, controlled, phase 3 trial. Lancet Oncol 22 (5): 643-654, 2021.33857412
Eggermont AM, Chiarion-Sileni V, Grob JJ, et al.: Adjuvant ipilimumab versus placebo after complete resection of high-risk stage III melanoma (EORTC 18071): a randomised, double-blind, phase 3 trial. Lancet Oncol 16 (5): 522-30, 2015.25840693
Dummer R, Hauschild A, Santinami M, et al.: Five-Year Analysis of Adjuvant Dabrafenib plus Trametinib in Stage III Melanoma. N Engl J Med 383 (12): 1139-1148, 2020.32877599
Long GV, Hauschild A, Santinami M, et al.: Final Results for Adjuvant Dabrafenib plus Trametinib in Stage III Melanoma. N Engl J Med 391 (18): 1709-1720, 2024.38899716

## Treatment of Unresectable Stage III, Stage IV, and Recurrent Melanoma

### Treatment Options for Unresectable Stage III, Stage IV, and Recurrent Melanoma

Treatment options for unresectable stage III, stage IV, and recurrent melanoma include the following:

1. Immunotherapy.
  a. Checkpoint inhibitors.
    - Anti–programmed cell death-1 (PD-1) and programmed death-ligand 1 (PD-L1) therapy.
      - Pembrolizumab.
      - Nivolumab.
    - Anti–cytotoxic T-lymphocyte antigen-4 (CTLA-4) therapy.
      - Ipilimumab.
  b. High-dose interleukin-2 (IL-2).
  c. Dual checkpoint inhibition.
    - CTLA-4 inhibitor plus PD-1 inhibitor.
    - LAG-3 inhibitor plus PD-1 inhibitor.
2. Signal transduction inhibitors.
  a. BRAF inhibitors (for patients who test positive for the BRAF V600 pathogenic variant).
    - Vemurafenib.
    - Dabrafenib.
  b. Mitogen-activated protein kinase (MEK) inhibitors.
    - Trametinib.
    - Cobimetinib.
  c. KIT inhibitors.
  d. Combination therapy with signal transduction inhibitors.
    - BRAF inhibitor plus MEK inhibitors.
      - Dabrafenib plus trametinib.
      - Vemurafenib plus cobimetinib.
      - Encorafenib plus binimetinib.
  e. Combination signal transduction inhibitor therapy plus PD-L1 inhibitor.
    - Cobimetinib and vemurafenib plus atezolizumab.
3. Tumor-infiltrating lymphocyte (TIL) therapy.
  a. Lifileucel.
4. Intralesional therapy.
  a. Talimogene laherparepvec (T-VEC).
5. Adjunctive local/regional therapy including surgical resection.
  a. Isolated limb infusion (ILI).
6. Palliative therapy.
  a. Chemotherapy.
  b. Radiation therapy.
7. Targeted therapy with single agents or combination therapy (under clinical evaluation).
8. Combinations of immunotherapy and targeted therapy (under clinical evaluation).
9. Intralesional injections (e.g., oncolytic viruses) (under clinical evaluation).
10. Complete surgical resection of all known disease versus best medical therapy (under clinical evaluation).
11. Isolated limb perfusion for unresectable extremity melanoma (under clinical evaluation).
12. Systemic therapy for unresectable disease (under clinical evaluation).

Two approaches—checkpoint inhibition and targeting the mitogen-activated protein kinase (MAPK) pathway—improved progression-free survival (PFS) and overall survival (OS) in randomized trials. Anti–PD-1 monotherapy (pembrolizumab or nivolumab) improved efficacy outcomes with better safety profiles when compared with treatment using single-agent anti–CTLA-4 (ipilimumab) or investigator choice of chemotherapy. The combination of anti–PD-1 and anti–CTLA-4 immunotherapies (nivolumab and ipilimumab) also prolongs PFS and OS compared with ipilimumab, but the combination is associated with significant toxicity. The efficacy seen with immunotherapy is independent of BRAF variant status.

Combinations of BRAF and MEK inhibitors have consistently shown superior efficacy compared with BRAF monotherapy. Improved PFS was seen when a PD-L1 inhibitor (atezolizumab) was added to the combination of a BRAF plus MEK inhibitor (vemurafenib plus cobimetinib); however, data on OS are immature. Further questions remain regarding triplet therapy, including how it compares with monotherapy checkpoint inhibition and if the concurrent administration is superior to sequential therapy (NCT02224781 (https://www.cancer.gov/clinicaltrials/NCT02224781)).

Because of the rapid development of new agents, combinations, and remaining questions, patients and their physicians are encouraged to consider a clinical trial for initial treatment and at the time of progression. Ongoing clinical trials address the following issues:

- The value of sequencing therapies, such as immunotherapy and targeted therapy.
- Optimal doses of combination immunotherapy to decrease toxicity and preserve efficacy.
- How to select the patients who will benefit from combination immunotherapy versus monotherapy.
- The role of PD-L1 expression as a biomarker for efficacy.
- The role of maintenance therapy.

#### Immunotherapy

##### Checkpoint inhibitors

###### Anti–PD-1 and PD-L1 therapy

The PD-1 pathway is a key immunoinhibitory mediator of T-cell exhaustion. Blockade of this pathway can lead to T-cell activation, expansion, and enhanced effector functions. PD-1 has two ligands, PD-L1 and PD-L2. The U.S. Food and Drug Administration (FDA) has approved two anti–PD-1 antibodies, pembrolizumab and nivolumab, based on improved OS in randomized trials.

###### Pembrolizumab

Evidence (pembrolizumab):

1. Previously treated patients. One study included 173 patients with unresectable or metastatic melanoma with disease progression within 24 weeks of the last dose of ipilimumab. If the patient had a BRAF V600 pathogenic variant, previous treatment with a BRAF inhibitor was also required. Patients were randomly assigned to one of two doses of pembrolizumab—2 mg/kg or 10 mg/kg—every 3 weeks. The trial excluded patients with an autoimmune disease, a condition requiring immunosuppression, or a history of severe immune-related adverse events (irAEs) from treatment with ipilimumab.
  - The median age was 61 years; 60% were male; 67% had an Eastern Cooperative Oncology Group (ECOG) performance status (PS) score of 0, and 33% had an ECOG PS of 1. Eighteen percent of patients had BRAF V600 pathogenic variants, 39% had an elevated lactate dehydrogenase (LDH) level, 64% had M1c disease, 9% had brain metastases, and 72% had undergone two or more therapies for advanced disease. The primary outcome measure was overall response rate according to Response Evaluation Criteria In Solid Tumors (RECIST, version 1.1) criteria as assessed by blinded independent central review.[1][Level of evidence B3]
  - The overall response rate was 26% (95% confidence interval [CI], -14 to 13; P = .96) for patients who received the 2 mg/kg dose, consisting of one complete response and 20 partial responses in 81 patients. Median follow-up was 8 months, and all patients had a minimum of 6 months of follow-up. Among the 21 patients with an objective response, 18 had ongoing responses, ranging from 1.4+ months to 8.5+ months.
  - Patients who received the 10 mg/kg dose had a similar response rate (26%), consisting of 20 responses in 76 patients. Responses were seen in patients with and without BRAF V600 pathogenic variants.
  - The approved dose was 2 mg/kg given as an intravenous (IV) infusion for 30 minutes every 3 weeks.
  Pembrolizumab was discontinued because of adverse events in 7% of the patients treated with 2 mg/kg, with 3% considered drug-related adverse events by the investigators. The most common adverse events were the following (2 mg/kg vs. 10 mg/kg arms):
  - Fatigue (33% vs. 37%).
  - Pruritus (23% vs. 19%).
  - Rash (18% vs. 18%).
  Other common adverse events included cough, nausea, decreased appetite, constipation, arthralgia, and diarrhea. The most frequent and serious adverse events that occurred in more than 2% of the 411 patients treated with pembrolizumab included renal failure, dyspnea, pneumonia, and cellulitis. Additional clinically significant irAEs included pneumonitis, colitis, hypophysitis, hyperthyroidism, hypothyroidism, nephritis, and hepatitis.
  The FDA label (http://www.accessdata.fda.gov/drugsatfda_docs/label/2014/125514lbl.pdf) provides recommendations for suspected irAEs, including withholding the drug and administering corticosteroids.
2. Previously untreated and treated patients. A multicenter international trial (KEYNOTE 006 (https://www.cancer.gov/clinicaltrials/NCT01866319) [NCT01866319]) randomly assigned 834 patients with metastatic melanoma in a 1:1:1 ratio to receive pembrolizumab (10 mg/kg IV every 2 weeks or every 3 weeks) or four cycles of ipilimumab (3 mg/kg every 3 weeks).[2] Patients were stratified by ECOG PS (0 vs. 1), line of therapy (first-line vs. second-line), and PD-L1 expression (positive vs. negative). The primary end points were PFS and OS.[2][Level of evidence A1]
  Approximately 66% of patients had received no previous systemic therapy for advanced melanoma. BRAF V600 pathogenic variants were present in 36% of patients and of these, approximately 50% had received previous BRAF inhibitor treatments. The study did not enroll patients with BRAF V600 pathogenic variants with high LDH levels and symptomatic or rapidly progressive disease who had not received anti-BRAF therapy, which could provide rapid clinical benefit. Approximately 80% of patients had PD-L1–positive tissue samples.
  - The final protocol-specified analysis of OS was conducted at a median follow-up of 23 months. Median OS was not reached in either pembrolizumab group; however, OS was 16.0 months for the ipilimumab group (hazard ratio [HR], 0.68; 95% CI, 0.53−0.87 for pembrolizumab every 2 weeks vs. ipilimumab; P = .0009 and 0.68; 95% CI, 0.53−0.86 for pembrolizumab every 3 weeks vs. ipilimumab; P = .0008). The 24-month survival rate was 55% in the groups who received pembrolizumab every 2 weeks and every 3 weeks compared with 43% in the ipilimumab group.[3]
  - Benefit was seen across all subgroups except for patients with PD-L1–negative tumors. However, since this subset was small (18% of patients) and the CI was wide, no definitive conclusions could be drawn from this study.

###### Nivolumab

Evidence (nivolumab):

1. Previously treated patients. Accelerated approval was based on a planned noncomparative interim analysis of the first 120 patients who received nivolumab with at least 6 months of follow-up from a multicenter, open-label trial (CheckMate 037 (https://www.cancer.gov/clinicaltrials/NCT01721746) [NCT01721746]). In this trial, patients were randomly assigned (2:1) to receive either nivolumab (3 mg/kg every 2 weeks) or the investigator’s choice of chemotherapy (either dacarbazine 1,000 mg/m^2^ IV every 3 weeks or the combination of carboplatin [area under the curve 6] every 3 weeks plus paclitaxel 175 mg/m^2^ every 3 weeks).[FDA label (http://www.accessdata.fda.gov/drugsatfda_docs/label/2014/125554lbl.pdf)][Level of evidence C3] Patients were required to have unresectable or metastatic melanoma that had progressed after treatment with ipilimumab. If the patient had a BRAF V600 pathogenic variant, previous treatment with a BRAF inhibitor was also required. The trial excluded patients with an autoimmune disease, a condition requiring immunosuppression, or a history of severe irAEs from treatment with ipilimumab.
  - The median age of patients was 58 years; 65% of patients were male; and ECOG PS was 0 in 58% of patients. BRAF V600 pathogenic variants were present in 22% of patients; 76% had M1c disease; 56% had elevated LDH levels; 18% had a history of brain metastases; and, 68% had previously received two or more systemic therapies for metastatic disease.
  - Objective response rate and OS were coprimary end points. The objective response rate was 32% (95% CI, 23%–41%), with four complete responses and 34 partial responses as assessed by RECIST 1.1 criteria and an independent central review. Among the 38 patients with responses, 33 (87%) had ongoing responses, with durations from 2.6+ to 10.0+ months.
  - Responses were seen in patients with and without BRAF V600 pathogenic variants.
  - Safety analysis is based on 268 patients. Nivolumab was discontinued because of adverse events in 9% of patients. Serious adverse events occurred in 41% of patients, and grade 3 and grade 4 adverse events occurred in 42% of patients. The most common adverse events were rash, cough, upper respiratory tract infection, and peripheral edema. Other important adverse events included ventricular arrhythmia, iridocyclitis, increased amylase and lipase, dizziness, and neuropathy.
  The FDA label provides recommendations for suspected irAEs, including withholding the drug and administering corticosteroids.
2. Previously untreated patients. A double-blind multicenter trial (CheckMate 066 (https://www.cancer.gov/clinicaltrials/NCT01721772) [NCT01721772]) included 418 patients with unresectable stage III or stage IV melanoma without BRAF pathogenic variants. Patients were randomly assigned (1:1) to receive either nivolumab (3 mg/kg every 2 weeks) and a dacarbazine-matched placebo (every 3 weeks) or dacarbazine (1,000 mg/m^2^ every 3 weeks with a nivolumab-matched placebo every 2 weeks). The primary end point was OS.[4][Level of evidence A1] The trial was conducted in 80 centers in Europe, Israel, Australia, Canada, and South America, which are countries where dacarbazine had been a standard first-line treatment in patients without BRAF pathogenic variants.
  - The Data and Monitoring Safety Board (DMSB) noted a potential difference in OS during safety review. In 2014, an abbreviated report from an unplanned interim–database lock was reviewed showing a significant difference in OS, in favor of nivolumab. The DMSB recommended that the study be unblinded and allow patients on dacarbazine to receive nivolumab. The intended sample size was approximately 410 patients; a total of 418 patients had been entered.
  - Results from the double-blind portion of the study before the crossover amendment showed that median OS was not reached in the nivolumab group and was 10.8 months (95% CI, 9.3–12.1) in the dacarbazine group. The 1-year OS rate was 72.9% (95% CI, 65.%–78.9%) in the nivolumab group and 42.1% (95% CI, 33.0%–50.9%) in the dacarbazine group. The HR_death_ was 0.42 (99.79% CI, 0.25–0.73; P < .001).
  - The most common adverse events in the nivolumab group were fatigue (19.9%), pruritus (17%), nausea (16.5%), and diarrhea (16%). Adverse events led to treatment discontinuation in 6.8% of patients in the nivolumab group and 11.7% of patients in the dacarbazine group. Adverse events with potential immunological etiology that occurred included gastrointestinal, hepatic, pulmonary, renal, endocrine, and skin. However, most resolved with a delay in study treatment, glucocorticoid administration, or both per management guidelines for nivolumab. No deaths were attributed to drug-related adverse events in either group.
3. Change in dosing regimen for nivolumab in metastatic melanoma.
  - In a population pharmacokinetic response analysis and a dose/exposure-response analysis, the flat dose of 240 mg of nivolumab every 2 weeks was considered pharmacokinetically equivalent to the dosing regimen of 3 mg/kg. Clinical safety and efficacy at the two doses appeared similar across body weight and tumor types in melanoma, non-small cell lung cancer, and renal cell carcinoma.[5]
  - The dosing regimen approved by the FDA for monotherapy has changed from 3 mg/kg to 240 mg IV every 2 weeks until disease progression or intolerable toxicity. The dosing regimen of 1 mg/kg of IV nivolumab when combined with ipilimumab will remain unchanged until after therapy with ipilimumab is complete, when the regimen will change to a 240 mg dose every 2 weeks until disease progression or intolerable toxicity.

###### Anti–cytotoxic T-lymphocyte antigen-4 (CTLA-4) therapy

###### Ipilimumab

Ipilimumab is a human monoclonal antibody that binds to CTLA-4, thereby blocking its ability to downregulate T-cell activation, proliferation, and effector function.

Approved by the FDA in 2011, ipilimumab has demonstrated clinical benefit by prolonging OS in randomized trials. Two prospective, randomized, international trials, one each in previously untreated and treated patients, supported the use of ipilimumab.[6,7]

Evidence (ipilimumab):

1. Previously treated patients. A total of 676 patients with previously treated, unresectable stage III or stage IV disease, and who were HLA-A*0201-positive, were enrolled in a three-arm, multinational, randomized (3:1:1), double-blind, double-placebo trial. A total of 403 patients were randomly assigned to receive ipilimumab (3 mg/kg every 3 weeks for 4 doses) with glycoprotein 100 (gp100) peptide vaccine. One hundred thirty-seven patients received ipilimumab (3 mg/kg every 3 weeks for 4 doses), and 136 patients received the gp100 vaccine. Patients were stratified by baseline metastases and previous receipt or nonreceipt of IL-2 therapy. Eighty-two of the patients had metastases to the brain at baseline.[7][Level of evidence A1]
  - The median OS was 10 months in patients who received ipilimumab alone and 10.1 months in those who received ipilimumab with the gp100 vaccine, compared with 6.4 months for patients who received the vaccine alone (HR of ipilimumab alone vs. gp100 alone, 0.66; P < .003; HR of ipilimumab plus vaccine vs. gp100 alone, 0.68; P < .001).
  - An analysis at 1 year showed that 44% of patients who were treated with ipilimumab and 45% of those treated with ipilimumab and the vaccine were alive, compared with 25% of the patients who received the vaccine only.
  - Grade 3 or grade 4 irAEs occurred in 10% to 15% of patients treated with ipilimumab. These irAEs most often included diarrhea or colitis, and endocrine-related events (e.g., inflammation of the pituitary). These events required cessation of therapy and institution of anti-inflammatory agents such as corticosteroids or, in four cases, infliximab (an antitumor necrosis factor-alpha antibody).
  - There were 14 drug-related deaths (2.1%), and seven deaths were associated with irAEs.
2. Previously untreated patients. A multicenter, international trial included 502 patients who were untreated for metastatic disease (adjuvant treatment was allowed). Patients were randomly assigned (1:1) to receive either ipilimumab (10 mg/kg) plus dacarbazine (850 mg/m^2^) or placebo plus dacarbazine (850 mg/m^2^) at weeks 1, 4, 7, and 10 followed by dacarbazine alone every 3 weeks through week 22. Patients with stable disease or an objective response and no dose-limiting toxic effects received ipilimumab or placebo every 12 weeks thereafter as maintenance therapy. The primary end point was survival. Patients were stratified according to ECOG PS and metastatic stage. Approximately 70% of the patients had an ECOG PS of 0, and the remainder of the patients had an ECOG PS of 1. Approximately 55% of patients had stage M1c disease.[6][Level of evidence A1]
  - The median OS was 11.2 months (95% CI, 9.4–13.6) in the ipilimumab-dacarbazine group versus 9.1 months (95% CI, 7.8–10.5) in the placebo-dacarbazine group. In the ipilimumab-dacarbazine group, estimated survival rates were 47.3% at 1 year, 28.5% at 2 years, and 20.8% at 3 years (HR_death_, 0.72; P < .001). In the placebo-dacarbazine group, the survival rates were 36.3% at 1 year, 17.9% at 2 years, and 12.2% at 3 years.
  - The most common study-drug–related adverse events were those classified as immune related. Grade 3 or grade 4 irAEs were seen in 38.1% of patients treated with ipilimumab plus dacarbazine versus 4.4% of patients treated with placebo plus dacarbazine. The most common events were hepatitis and enterocolitis.
  - No drug-related deaths occurred.

Clinicians and patients should be aware that immune-mediated adverse reactions may be severe or fatal. Early identification and treatment are necessary, including potential administration of systemic glucocorticoids or other immunosuppressants according to the immune-mediated adverse reaction management guide provided by the manufacturer.[8]

##### High-dose IL-2

The FDA approved IL-2 in 1998 because of durable complete responses in eight phase I and II studies. Phase III trials comparing high-dose IL-2 to other re-treatments, providing an assessment of relative impact on OS, have not been conducted.

Evidence (high-dose IL-2):

1. Based on a pooled analysis of 270 patients from eight single- and multi-institutional trials in 22 institutions conducted between 1985 and 1993, results included:
  - High-dose IL-2 demonstrated a complete response rate of 6% to 7%.[9]
  - With a median follow-up time for surviving patients of at least 7 years, the median duration of complete responses was not reached but was at least 59 months.[10]

Strategies to improve this therapy are an active area of investigation.

##### Dual checkpoint inhibition

T cells coexpress several receptors that inhibit T-cell function. Preclinical data and early clinical data suggest that co-blockade of two inhibitory receptors may be more effective than blockade of either alone.[11] This led to a phase III trial (NCT01844505 (https://www.cancer.gov/clinicaltrials/NCT01844505)) comparing each single agent with the combination of ipilimumab and nivolumab, and another phase III trial comparing nivolumab to the combination of nivolumab and relatlimab (NCT03470922 (https://www.cancer.gov/clinicaltrials/NCT03470922)). The FDA has approved both the ipilimumab-nivolumab and the nivolumab-relatlimab combinations.

###### CTLA-4 inhibitor plus PD-1 inhibitor

Evidence (ipilimumab plus nivolumab):

1. Previously untreated patients. In an international double-blind trial (CheckMate 067), 945 previously untreated patients with unresectable stage III or IV melanoma were randomly assigned in a 1:1:1 ratio to receive one of the following regimens:
  - Arm 1: nivolumab (3 mg/kg every 2 weeks) plus placebo;
  - Arm 2: nivolumab (1 mg/kg every 3 weeks) plus ipilimumab (3 mg/kg every 3 weeks for 4 doses) followed by nivolumab (3 mg/kg every 2 weeks for cycle 3 and beyond); or
  - Arm 3: ipilimumab (3 mg/kg every 3 weeks for 4 doses) plus placebo.
  PFS and OS were coprimary end points. The study was powered to compare the combination of nivolumab plus ipilimumab with ipilimumab monotherapy, and nivolumab monotherapy with ipilimumab monotherapy. The study was not powered to compare combination ipilimumab plus nivolumab with nivolumab.
  Patients were stratified according to tumor PD-L1 status assessed in a central laboratory by immunohistochemical testing (positive vs. negative or indeterminate), BRAF pathogenic variant status (V600 variant−positive vs. wild-type), and American Joint Committee on Cancer stage. Characteristics at baseline were as follows: 74% of patients had an ECOG PS of 0; 36% had elevated LDH levels; 31.5% had BRAF pathogenic variants; and 58% had M1c disease. A minority of patients (23.6%) had PD-L1–positive tumors.[12][Level of evidence A1]
  a. The prospectively defined coprimary analysis of PFS occurred after all patients had at least 9 months of follow-up. Treatment with nivolumab alone or in combination with ipilimumab resulted in significantly longer PFS than with ipilimumab alone. Results were consistent across the prespecified stratification factors. Median PFS was 6.9 months (95% CI, 4.3–9.5) with nivolumab, 11.5 months (95% CI, 8.9–16.7) with nivolumab plus ipilimumab, and 2.9 months (95% CI, 2.8–3.4) with ipilimumab.
  b. The prospectively specified coprimary analysis of OS was to occur at 28 months. With 467 deaths, the OS rate at this time point was 59% in the nivolumab group, 64% in the combination group, and 45% in the ipilimumab group (HR_death_ for the combination vs. ipilimumab, 0.55 [98% CI, 0.42–0.72; P< .001]; HR_death_ with nivolumab vs. ipilimumab 0.63 [98% CI, 0.48–0.81; P< .001]).[13]
  c. In a descriptive analysis with a minimum follow-up of 36 months, the following data were found:
    - OS rates were 52% in the nivolumab group, 58% in the combination group, and 34% in the ipilimumab group.
    - The median OS was not reached in the combination arm (95% CI, 38.2 months–not reached). Median OS in the single-agent nivolumab and ipilimumab groups were 37.6 months (95% CI, 29.1–not reached) and 19.9 months (95% CI, 16.9–24.6), respectively.
    - For the combination versus ipilimumab, the HR_death_ was 0.55 (99.5% CI, 0.45–0.69; P < .001); for nivolumab versus ipilimumab, the HR was 0.65 (99.5% CI, 0.53–0.80; P < .001).
  d. Adverse events were highest in the combination arm and need to be monitored carefully. Grades 3 to 4 treatment-related adverse events occurred in 16.3% of patients in the nivolumab group, 27.3% of patients in the ipilimumab group, and 55% of patients in the combination group. The most frequent reason for treatment discontinuation was disease progression in the two monotherapy arms—49% with nivolumab and 65% with ipilimumab. The most frequent reason for discontinuation in the combination group was toxicity (38%).
  e. Four therapy-related deaths were reported, which were attributed to neutropenia (nivolumab group), colon perforation (ipilimumab group), liver necrosis, and autoimmune myocarditis (combination ipilimumab and nivolumab).
  f. Analyses of PD-L1 expression level associated with OS at 3 years showed that expression levels alone are not a reliable predictor of OS.
  g. In a final analysis with a minimum follow-up of 10 years, the following data were reported:
    - The 10-year OS rate was 34% in the combination group, 26% in the nivolumab group, and 16% in the ipilimumab group.
    - The median OS was 71.9 months (95% CI, 51.6–not reached) in the combination group, 36.9 months (95% CI, 30.7–46.6) in the nivolumab group, and 19.9 months (95% CI, 16.8–24.6) in the ipilimumab group.
    - HR_death_, compared with the ipilimumab group, was 0.53 (95% CI, 0.44–0.65) for the combination group and 0.70 (95% CI, 0.59–0.84) for the nivolumab group.[14]
2. Melanoma metastatic to the brain. Patients with at least one measurable, nonirradiated brain metastasis were eligible for treatment with systemic dual immunotherapy in an open-label, multicenter phase II trial (CheckMate 204 (https://www.cancer.gov/clinicaltrials/NCT02320058) [NCT02320058]).[15][Level of evidence C3] Eligibility required no need for immediate intervention, an absence of neurological signs or symptoms, and no glucocorticoids within 14 days of study treatment. Patients may have received previous stereotactic radiosurgery or excision of up to three brain metastases. Positive PD-L1 expression was not required.
  Treatment consisted of nivolumab (1 mg/kg) plus ipilimumab (3 mg/kg) every 3 weeks for up to 4 doses, followed by nivolumab (3 mg/kg) every 2 weeks until progression or unacceptable toxicity.
  The primary end point was rate of intracranial clinical benefit assessed by the investigator per RECIST criteria and defined as the percentage of patients with a complete response, partial response, or stable disease for at least 6 months. A total of 28 sites in the United States enrolled 101 patients, 94 of whom had a minimum follow-up of 6 months; the data on that population are reported below.
  - Clinical benefit (in the brain) was seen in 57% of patients (95% CI, 47%–68%); 24 patients (26%) had a complete response, 28 patients (30%) had a partial response, and 2 patients (2%) had stable disease that lasted for 6 months or longer. Similar rates of objective response (50%) were seen in patients with extracranial lesions, although fewer patients had a complete response (7%).
  - A subgroup analysis indicated responses in both PD-L1–positive and PD-L1–negative patients (baseline status not known in 20/94 patients).
  - The median follow-up of the 94 patients was 14 months. Median time to intracranial response was 2.3 months (range, 1.1−10.8), and time to extracranial response was 2.1 months (range, 1.1−15.0).
  - The most common treatment-related adverse event of any grade in the nervous system was headache (21 patients [22%]), with 3 patients (3%) having headaches of grade 3 or 4. Other treatment-related neurological adverse events of grade 3 or 4 were brain edema (2 patients [2%]), intracranial hemorrhage (1 patient [1%]), peripheral motor neuropathy (1 patient [1%]), and syncope (1 patient [1%]). Each of these adverse events led to treatment discontinuation, and the one reported case of peripheral motor neuropathy was irreversible. The investigator determined one death to be related to the study treatment (grade 5 immune-related myocarditis).
  - Progression was documented in 33 patients (35%); 17 patients (18%) had intracranial progression only, 4 patients (4%) had extracranial progression only, and 12 patients (13%) had progression in both intracranial and extracranial sites.

###### LAG-3 inhibitor plus PD-1 inhibitor

Evidence (relatlimab plus nivolumab):

1. A multinational, phase II/III, double-blind trial (RELATIVITY-047 (https://www.cancer.gov/clinicaltrials/NCT03470922) [NCT03470922]) included 714 patients with previously untreated, histologically confirmed, unresectable stage III or IV melanoma. Patients were randomly assigned in a 1:1 ratio to receive either 160 mg of relatlimab and 480 mg of nivolumab in a fixed-dose combination (n = 355) or 480 mg of nivolumab (n = 359). The characteristics of the patients at baseline were well balanced between the treatment groups. Both therapies were given in a single 60-minute IV infusion every 4 weeks. The primary end point was PFS assessed according to RECIST, version 1.1. Secondary end points included OS and objective response. Patients who had received previous adjuvant or neoadjuvant therapies containing a PD-1, CTLA-4, BRAF, or MEK inhibitor (or a combination of BRAF and MEK inhibitors) were eligible if the therapy was completed at least 6 months before the date of recurrence. Key exclusion criteria were uveal melanoma and active, untreated brain or leptomeningeal metastases.[16]
  - The median PFS was 10.1 months (95% CI, 6.4–15.7) in the relatlimab-nivolumab group and 4.6 months (95% CI, 3.4–5.6) in the nivolumab-alone group (HR_progression or death_, 0.75; 95% CI, 0.62–0.92; P = .006). The 12-month PFS rate was 47.7% (95% CI, 41.8%–53.2%) in the relatlimab-nivolumab group and 36.0% (95% CI, 30.5%–41.6%) in the nivolumab-alone group.[16][Level of evidence B1]
  - Grade 3 or 4 treatment-related adverse events occurred in 18.9% of the patients in the relatlimab-nivolumab group and 9.7% of patients in the nivolumab-alone group. Treatment-related adverse events led to treatment discontinuation in 14.6% of patients in the relatlimab-nivolumab group and 6.7% of patients in the nivolumab-alone group. The most common categories of immune-mediated adverse events that occurred in the relatlimab-nivolumab group were hypothyroidism or thyroiditis (18.0%), rash (9.3%), and diarrhea or colitis (6.8%). Myocarditis occurred in 1.7% of the patients in the relatlimab-nivolumab group and 0.6% of patients in the nivolumab-alone group.
  - The relatlimab-nivolumab combination was beneficial compared with nivolumab alone, regardless of LAG-3 expression or BRAF pathogenic variant status. OS and response rate data have not been reported.

#### Signal transduction inhibitors

Studies indicate that both BRAF and MEK inhibitors, as single agents and in combination, can significantly impact the natural history of melanoma, although they do not appear to provide a cure.

##### BRAF inhibitors

Treatment with BRAF inhibitors is discouraged for patients with wild-type BRAF melanoma because data from preclinical models have demonstrated that BRAF inhibitors can enhance rather than downregulate the MAPK pathway in tumor cells with wild-type BRAF and upstream RAS pathogenic variants.[17-20]

###### Vemurafenib

Vemurafenib is an orally available, small-molecule, selective BRAF kinase inhibitor that was approved by the FDA in 2011 for patients with unresectable or metastatic melanoma and BRAF V600E pathogenic variants.

Evidence (vemurafenib):

1. Previously untreated patients. The approval of vemurafenib was supported by an international multicenter trial (BRIM-3 (https://www.cancer.gov/clinicaltrials/NCT01006980) [NCT01006980]) that screened 2,107 patients with previously untreated stage IIIC or IV melanoma for BRAF V600 pathogenic variants and identified 675 patients via the cobas 4800 BRAF V600 Mutation Test.[21] Patients were randomly assigned to receive either vemurafenib (960 mg by mouth twice a day) or dacarbazine (1,000 mg/m^2^ IV every 3 weeks). Coprimary end points were rates of OS and PFS. At the planned interim analysis, the DMSB determined that both the OS and PFS end points had met the prespecified criteria for statistical significance in favor of vemurafenib and recommended that patients in the dacarbazine group be allowed to cross over to receive vemurafenib.[21][Levels of evidence A1 and B1]
  - A total of 675 patients were evaluated for OS. Although the median survival had not yet been reached for vemurafenib and the data were immature for reliable Kaplan-Meier estimates of survival curves, the OS in the vemurafenib arm was clearly superior to that in the dacarbazine arm.
  - The HR_death_ in the vemurafenib group was 0.37 (95% CI, 0.26–0.55; P < .001). The survival benefit in the vemurafenib group was observed in each prespecified subgroup, for example, age, sex, ECOG PS, tumor stage, LDH level, and geographical region.
  - The HR for tumor progression was 0.26 (95% CI, 0.20–0.33; P < .001) in the vemurafenib arm. The estimated median PFS was 5.3 months in the vemurafenib arm versus 1.6 months in the dacarbazine arm.
  - Twenty patients had non-BRAF V600E pathogenic variants: 19 with BRAF V600K and 1 with BRAF V600D. Four patients with BRAF V600K pathogenic variants had a response to vemurafenib.
  - Adverse events required dose modification or interruption in 38% of patients who received vemurafenib and 16% of those who received dacarbazine. The most common adverse events with vemurafenib were cutaneous events, arthralgia, and fatigue. Cutaneous squamous cell carcinoma (SCC), keratoacanthoma, or both developed in 18% of patients and were treated by simple excision. The most common adverse events with dacarbazine were fatigue, nausea, vomiting, and neutropenia. For more information, visit Fatigue and Nausea and Vomiting Related to Cancer Treatment.
2. Previously treated patients. A multicenter phase II trial included 132 patients with BRAF V600E or BRAF V600K pathogenic variants. Patients received vemurafenib (960 mg by mouth twice a day). Of the enrolled patients, 61% had stage M1c disease, and 49% had an elevated LDH level. All patients had received one or more previous therapies for advanced disease. Median follow-up was 12.9 months.[22][Level of evidence C3]
  - An independent review committee (IRC) reported a response rate of 53% (95% CI, 44%–62%), with eight patients (6%) achieving a complete response.
  - Median duration of response per IRC assessment was 6.7 months (95% CI, 5.6–8.6). Most responses were evident at the first radiological assessment at 6 weeks. However, some patients did not respond until after receiving therapy for more than 6 months.

###### Dabrafenib

Dabrafenib is an orally available, small-molecule, selective BRAF inhibitor that was approved by the FDA in 2013. It is used for the treatment of patients with unresectable or metastatic melanoma and BRAF V600E pathogenic variants as detected by an FDA-approved test. Dabrafenib and other BRAF inhibitors are not recommended for the treatment of BRAF wild-type melanomas, as in vitro experiments suggest there may be a paradoxical stimulation of MAPK signaling resulting in tumor promotion.

Evidence (dabrafenib):

1. An international multicenter trial (BREAK-3 (https://www.cancer.gov/clinicaltrials/NCT01227889) [NCT01227889]) compared dabrafenib with dacarbazine. A total of 250 patients with unresectable stage III or IV melanoma and BRAF V600E pathogenic variants were randomly assigned in a 3:1 ratio to receive dabrafenib (150 mg by mouth daily) or dacarbazine (1,000 mg/m^2^ IV every 3 weeks). IL-2 was allowed as a previous treatment for advanced disease. The primary end point was PFS; patients could cross over at the time of progressive disease after confirmation by a blinded IRC.[23][Level of evidence B1]
  - With 126 events, the HR for PFS was 0.30 (95% CI, 0.18–0.51; P < .0001). The estimated median PFS was 5.1 months for dabrafenib versus 2.7 months for dacarbazine. OS data are limited by the median duration of follow-up and crossover. The partial response rate was 47% and the complete response rate was 3% in patients who received dabrafenib, compared with a partial response rate of 5% and a complete response rate of 2% for those who received dacarbazine.
  - The most frequent adverse events in patients treated with dabrafenib were cutaneous findings (i.e., hyperkeratosis, papillomas, palmar-plantar erythrodysesthesia), pyrexia, fatigue, headache, and arthralgia. Cutaneous SCC or keratoacanthoma occurred in 12 patients, basal cell carcinoma occurred in four patients, mycosis fungoides occurred in one patient, and new melanoma occurred in two patients.

##### MEK inhibitors

###### Trametinib

Trametinib is an orally available, small-molecule, selective inhibitor of MEK1 and MEK2. BRAF activates MEK1 and MEK2 proteins, which in turn, activate MAPK. Preclinical data suggest that MEK inhibitors can restrain growth and induce cell death of some BRAF-altered human melanoma tumors.

In 2013, the FDA approved trametinib for patients with unresectable or metastatic melanoma with BRAF V600E or V600K pathogenic variants, as determined by an FDA-approved test.

Evidence (trametinib):

1. A total of 1,022 patients were screened for BRAF pathogenic variants, resulting in 322 eligible patients (281 with BRAF V600E, 40 with BRAF V600K, and one with both variants).[24] One previous treatment (biological or chemotherapy) was allowed; however, no previous treatment with a BRAF or MEK inhibitor was permitted. Patients were randomly assigned in a 2:1 ratio to receive either trametinib (2 mg every day) or IV chemotherapy (either dacarbazine 1,000 mg/m^2^ every 3 weeks or paclitaxel 175 mg/m^2^ every 3 weeks). Crossover for patients randomly assigned to chemotherapy was allowed. The primary end point was PFS.
  - The investigator-assessed PFS was 4.8 months in patients who received trametinib and 1.5 months in patients who received chemotherapy (HR for PFS or death, 0.45; 95% CI, 0.33–0.63; P < .001). A radiology review blinded-to-treatment arm resulted in similar outcomes. Median OS has not been reached.
  - Adverse events leading to dose interruptions occurred in 35% of patients in the trametinib group and 22% of those in the chemotherapy group. Adverse events leading to dose reductions occurred in 27% of patients who received trametinib and in 10% of those who received chemotherapy.
  - The most common adverse events included rash, diarrhea, nausea, vomiting, fatigue, peripheral edema, alopecia, hypertension, and constipation. Cardiomyopathy (7%), interstitial lung disease (2.4%), central serous retinopathy (<1%), and retinal-vein occlusion (<1%) are uncommon but serious adverse events associated with trametinib. On-study cutaneous SCCs were not observed. For more information, visit Fatigue and Nausea and Vomiting Related to Cancer Treatment.

###### Cobimetinib

Cobimetinib is a small-molecule, selective MEK inhibitor that the FDA approved in 2015 for use in combination with the BRAF inhibitor vemurafenib. For more information, visit the Combination therapy with signal transduction inhibitors section.

##### KIT inhibitors

Early data suggest that mucosal or acral melanomas with activating pathogenic variants or amplifications in KIT may be sensitive to a variety of c-KIT inhibitors.[25-27] Phase II and phase III trials are available for patients with unresectable stage III or stage IV melanoma and KIT pathogenic variants.

##### Combination therapy with signal transduction inhibitors

Results from phase III trials comparing three different combinations of BRAF-MEK inhibitors with BRAF inhibitor monotherapy have consistently shown that combination therapy is superior to BRAF monotherapy.

Secondary resistance to BRAF inhibitor monotherapy in patients with BRAF V600 pathogenic variants may be associated with reactivation of the MAPK pathway. Therefore, combinations of signal transduction inhibitors that block different sites in the same pathway or sites in multiple pathways are an active area of research.

###### BRAF inhibitor plus MEK inhibitors

###### Dabrafenib plus trametinib

Evidence (dabrafenib plus trametinib):

1. Previously untreated. An international, double-blind, phase III trial (COMBI-d (https://www.cancer.gov/clinicaltrials/NCT01584648) [NCT01584648]) without crossover included 423 previously untreated patients with unresectable stage IIIC or stage IV melanoma and BRAF V600E or V600K pathogenic variants. Patients were randomly assigned to receive either the combination of dabrafenib (150 mg by mouth twice a day) plus trametinib (2 mg by mouth every day) or dabrafenib plus placebo. The primary end point was investigator-assessed PFS. The protocol included a prespecified interim analysis for OS at the time of analysis of the primary end point. Patients were stratified by baseline LDH levels and BRAF genotype.[28][Level of evidence B1]
  - Median PFS was 9.3 months for the combination versus 8.8 months for dabrafenib plus placebo. The HR_death_ or progression was 0.75 (95% CI, 0.57–0.99; P = .03). Updated data at the time of final analysis of OS revealed a median PFS of 11.0 months for the combination versus 8.8 months for dabrafenib plus placebo. The HR_PFS or death_ was 0.67 (95% CI, 0.53–0.84; P = .0004; unadjusted for multiple testing).[29]
  - A prespecified final analysis of OS was conducted at 70% of events. Median OS was 25.1 months in the dabrafenib-plus-trametinib group (66% of events) versus 18.7 months in the dabrafenib-plus-placebo group (76% of events). The HR was 0.71 (95% CI, 0.55–0.92; P = 0.01).
  - Permanent discontinuations of study drugs were reported in 9% of patients who received the combination and in 5% of patients treated with dabrafenib only.
  - The incidence of grade 3 to grade 4 adverse events was similar between the groups (35% with the combination and 37% with dabrafenib only). Pyrexia occurred more frequently with the combination and was treated with immediate temporary cessation of the study drug in either group; prophylactic glucocorticoids may prevent recurring episodes. Hyperproliferative cutaneous events, including cutaneous SCCs, were considered related to paradoxical activation of the MAPK pathway and occurred less frequently with the addition of the MEK inhibitor. Rare, but serious, adverse events included decreased ejection fraction and chorioretinopathy.
2. Previously untreated. An international, open-label, phase III trial (COMBI-v (https://www.cancer.gov/clinicaltrials/NCT01597908) [NCT01597908]) included 704 previously untreated patients with metastatic melanoma and BRAF V600 pathogenic variants. Patients were randomly assigned to receive standard doses of either the combination of dabrafenib plus trametinib or vemurafenib as first-line therapy. The primary end point was OS.[30][Level of evidence A1]
  - An interim analysis for OS was planned when 202 of the final 288 events occurred. Per protocol, the DMSB used adjusted efficacy boundaries for actual events (222) (2-sided P < .0214 for efficacy and P > .2210 for futility). The DMSB recommended stopping for efficacy, and the interim analysis is considered to be the final analysis of OS. A protocol amendment was issued to allow crossover to the combination therapy arm.
  - A total of 100 patients (28%) in the combination arm and 122 (35%) in the vemurafenib group had died (HR, 0.69; 95% CI, 0.53–0.89; P = .005). Median OS for patients treated with vemurafenib was 17.2 months; the median has not been reached in the combination therapy arm.
3. Previously untreated. A pooled analysis of the 563 patients who were randomly assigned to receive dabrafenib plus trametinib in the COMBI-d (double-blinded) and COMBI-v (open label) trials (described above) provides estimated 5-year outcomes.[31] After the study, 53% of patients received subsequent treatment; two-thirds of these patients received immunotherapy.
  - Sixty-three percent of patients died (64% in COMBI-d and 61% in COMBI-v) after a median follow-up of 22 months (range, 0−76 months).
  - The estimated 5-year OS rate was 34% (95% CI, 30%−38%), and the investigator-assessed PFS rate was 19% (95% CI, 15%−22%).
  - A complete response, which occurred in 109 patients (19%), was associated with an OS rate of 71% (95% CI, 62%−79%) at 5 years.

###### Vemurafenib plus cobimetinib

Evidence (vemurafenib plus cobimetinib):

1. Previously untreated. An international phase III trial included 495 patients with previously untreated, unresectable, stage IIIC or stage IV melanoma and BRAF V600 pathogenic variants. Patients were randomly assigned to receive either the combination of vemurafenib (960 mg by mouth every day) and cobimetinib (60 mg by mouth every day for 21 days followed by a 7-day rest period) or vemurafenib plus placebo. The primary end point was investigator-assessed PFS. Crossover at time of PFS was not allowed. Patients were stratified by stage and geographic region. Two interim analyses of OS were prespecified, with the first specified at the time of analysis of the primary end point.[32][Level of evidence B1]
  - The median PFS was 9.9 months in patients who received the combination versus 6.2 months in patients treated with vemurafenib plus placebo. The HR_progression or death_ was 0.51 (95% CI, 0.39–0.68; P = .001).
  - The first interim analysis of OS is immature because of the few events in both arms; therefore, median survival was not reached in either study group.
  - Rate of withdrawal of therapy caused by adverse events was similar between the groups (13% for patients treated with the combination and 12% for patients treated with vemurafenib only). Six deaths were attributed to adverse events in the combination group, and three deaths were attributed to adverse events in the vemurafenib-only group.
  - The incidence of grade 3 to grade 4 adverse events was similar between the groups (62% in patients treated with the combination and 58% in patients treated with vemurafenib alone). Rare, but serious, adverse events included chorioretinopathy, retinal detachment, decreased ejection fraction, and QT prolongation. Hyperproliferative cutaneous events, including cutaneous SCC, were considered to be related to paradoxical activation of the MAPK pathway and occurred less frequently with the addition of the MEK inhibitor.

###### Encorafenib plus binimetinib

Encorafenib is a small-molecule BRAF inhibitor, and binimetinib is a small-molecule MEK inhibitor. The combination of these two agents is approved for the treatment of unresectable or metastatic melanoma with BRAF V600E or V600K pathogenic variants, as detected by an FDA-approved test. The combination has demonstrated improved PFS and OS compared with vemurafenib. However, neither is approved as single-agent therapy.

Evidence (encorafenib plus binimetinib):

1. Previously untreated or progression on or after first-line immunotherapy. An international, open-label, phase III trial (COLUMBUS (https://www.cancer.gov/clinicaltrials/NCT01909453) [NCT01909453]) included 577 patients with stage IIIB, IIIC, or IV melanoma and BRAF V600 pathogenic variants. Patients were randomly assigned in a 1:1:1 ratio to receive encorafenib (450 mg every day) plus binimetinib (45 mg twice a day), encorafenib monotherapy (300 mg every day), or vemurafenib monotherapy (960 mg twice a day).[33,34] The primary end point was PFS for the combination versus vemurafenib alone as assessed by a blinded IRC with a secondary end point of OS.
  - Approximately 5% of patients had received previous checkpoint inhibitor therapy.
  - With a median follow-up of 16.6 months, the median PFS was 14.9 months (95% CI, 11.0–18.5) with the combination versus 7.3 months (95% CI, 5.6–8.2) with vemurafenib alone. The HR_progression or death_ was 0.54 (95% CI, 0.41–0.71; 2-sided P < .0001).
  - With a median follow-up of 36.8 months for the secondary end point of OS, the median OS was 33.6 months (95% CI, 24.4–39.2) for patients in the combination arm and 16.9 months (95% CI, 14.0–24.5) for patients treated with vemurafenib alone (HR, 0.61; 95% CI, 0.47–0.79; P < .0001). Subsequent treatments after discontinuation of the study drug were received by 42% of patients in the combination group and 62% of patients in the vemurafenib-alone group.[33,34][Level of evidence A1]
  - The incidence of grade 3 to 4 adverse events was 58% with combination therapy and 63% with vemurafenib alone. Serious adverse events occurred in 34% of the combination group and 37% of the vemurafenib-alone group. The most common adverse events in the combination group included gastrointestinal symptoms and elevation of gamma-glutamyl transferase (GGT), elevation of creatine phosphokinase (CPK), left ventricular dysfunction (8%), and serous retinopathy (20%), mostly grade 1 to 2 (monitoring guidelines are provided in the drug label). Patients who received vemurafenib had more pyrexia and cutaneous toxicities. Study drug discontinuations from adverse events occurred in 15% of patients in the combination group and 17% of patients in the vemurafenib-alone group. No deaths were related to treatment; however, one death from suicide occurred in the combination arm.

##### Combination signal transduction inhibitor therapy plus PD-L1 inhibitor

###### Cobimetinib and vemurafenib plus atezolizumab

Evidence (cobimetinib and vemurafenib plus atezolizumab):

1. A double-blind, placebo-controlled, multicenter trial (IMspire150 (https://www.cancer.gov/clinicaltrials/NCT02908672) [NCT02908672]) included 514 patients with unresectable stage IIIC or metastatic melanoma and BRAF V600 pathogenic variants. Patients were randomly assigned (1:1) to receive first-line therapy with cobimetinib plus vemurafenib with either atezolizumab or placebo.[35] Eligibility criteria included ECOG PS scores of 0 to 1, measurable disease, and no previous systemic treatment for metastatic melanoma. Patients with untreated or actively progressing brain metastases or a history of serious autoimmune disease were excluded. Previous adjuvant therapy was allowed (14% of patients).
  After all patients in both arms received a 28-day cycle of cobimetinib and vemurafenib, patients received atezolizumab (840 mg IV every 2 weeks) or placebo in addition to the combination BRAF-MEK inhibitor therapy. The primary efficacy end point was investigator-assessed PFS per RECIST 1.1 criteria.
  - At a median follow-up of 19 months, the primary investigator median PFS was 15 months (95% CI, 11.4−18.4) in the atezolizumab arm and 11 months (95% CI, 9.3−12.7) in the placebo arm (HR, 0.78; 95% CI, 0.63−0.97; P = .0249).
  - An IRC assessment of the triplet therapy found a PFS of 16 months (95% CI, 11.3−18.5), compared with 12 months in the control arm (95% CI, 10.8−14.7) (HR, 0.85; 95% CI, 0.67−1.07).
  - Objective response rates and complete responses were similar between the treatment groups.
  - Data are not mature for OS.
  - Serious adverse events and treatment discontinuations because of toxicity were similar between the arms. Grade 5 adverse events occurred in seven patients in each arm. Two patients with hepatic failure in the atezolizumab group and one patient with pulmonary hemorrhage in the control group were considered treatment related.

The impact of triplet therapy on OS, or when compared with checkpoint inhibitor monotherapy, or to sequential therapy with combination BRAF-MEK inhibitor therapy, preceded or followed by checkpoint inhibition (ongoing trial NCT02224781 (https://www.cancer.gov/clinicaltrials/NCT02224781)) is unknown.

#### Tumor-infiltrating lymphocyte (TIL) therapy

##### Lifileucel

Lifileucel is an autologous TIL therapy. The FDA approved lifileucel for the treatment of adult patients with unresectable or metastatic melanoma who have previously received a PD-1 blocking antibody and, if BRAF V600 variant–positive, a BRAF inhibitor with or without a MEK inhibitor.

Evidence (lifileucel):

1. A multicenter, multicohort, open-label trial (C-144-01 (https://www.cancer.gov/clinicaltrials/NCT02360579) [NCT02360579]) evaluated the efficacy and safety of lifileucel in patients with unresectable or metastatic melanoma. The pivotal cohort (cohort 4) included 73 adult patients who had received prior anti–PD-1 therapy and, if BRAF V600 variant–positive, a BRAF inhibitor with or without a MEK inhibitor. Most patients had also received prior ipilimumab. All patients had an ECOG performance status of 0 or 1.
  Patients underwent nonmyeloablative lymphodepleting chemotherapy followed by a single infusion of lifileucel and subsequent high-dose IL-2. Tumors were resected and processed to manufacture the autologous TIL product prior to lymphodepletion. Efficacy was assessed according to objective response rate and duration of response.[36][Level of evidence B4]
  - At a median follow-up of 27.6 months. the objective response rate was 31.5% (95% CI, 21.1%–43.4%), including 4 complete responses and 19 partial responses. The median duration of response was not reached, and 44% of responses lasted 12 months or longer.[36]
  - In a supporting pooled efficacy set that included 153 patients, the objective response rate was 31.4% (95% CI, 24.1%–39.4%). The median duration of response was not reached, with 54.2% of responses maintained at 12 months.
  - In a subsequent analysis of the pooled efficacy cohort at a median follow-up of 48.1 months, the median OS was 13.9 months. The 3-year and 4-year OS rates were 28.4% and 21.9%, respectively.[37]
  - The most common grade 3 or higher adverse events were associated with lymphodepleting chemotherapy and IL-2 administration, including thrombocytopenia, anemia, febrile neutropenia, and hypotension.
  - Treatment-related mortality was not observed, although high-grade toxicities required inpatient monitoring and supportive care. This is an intense regimen that may only be offered at tertiary centers with experience in its administration.

Lifileucel is given as a one-time treatment and is the first individualized TIL therapy approved for patients with advanced melanoma refractory to PD-1 blockade.

#### Intralesional therapy

##### Talimogene laherparepvec (T-VEC)

T-VEC is a genetically modified, herpes simplex virus type 1 (HSV1) oncolytic therapy approved for local intralesional injection into unresectable cutaneous, subcutaneous, and nodal lesions in patients with melanoma that recurs after initial surgery. T-VEC is designed to replicate within tumors, causing lysis, and to produce granulocyte-macrophage colony-stimulating factor (GM-CSF). Release of antigens together with virally derived GM-CSF may promote an antitumor immune response. However, the exact mechanism of action is unknown.

The approval of T-VEC by the FDA was based on data that demonstrated shrinkage of lesions. However, improvement of OS, an effect on visceral metastases, or improvement in quality of life has not been shown.

Evidence (T-VEC):

1. In a multinational open-label trial (NCT00769704 (https://www.cancer.gov/clinicaltrials/NCT00769704)), 436 patients were randomly assigned (2:1) to receive either intralesional T-VEC or subcutaneous GM-CSF for at least 6 months or until there were no more injectable lesions.[38][Level of evidence B3] Eligible patients had stage IIIB, IIIC, or IV melanoma with unresectable, bidimensionally measurable lesions. The primary end point was durable response rate (DRR) (complete response or partial response lasting for >6 months) as assessed by independent review. The study was stratified by site of first recurrence, presence of liver metastases, disease stage, and previous nonadjuvant systemic treatment.
  a. The median patient age was 63 years (range, 22–94), 70% of patients had a baseline ECOG PS score of 0, 30% had stage III disease, and 70% had stage IV disease (27% M1a; 21% M1b; and 22% M1c). Previous therapy for melanoma had been received by 53% of the patients.
  b. The first dose only was administered at 106 plaque-forming units (pfu)/mL to a maximum of 4 mL for all lesions combined. Subsequent doses were administered at 8 pfu/mL up to 4.0 mL for all injected lesions combined with the injected volume based on the size of the lesion. Injection into visceral lesions was not allowed.
  c. In patients treated with T-VEC, 16% (95% CI, 12.0%–20.5%) had a DRR versus 2% (95% CI, 0%–4.5%) in patients who received GM-CSF. Subgroup analysis suggested that the differences in DRRs between T-VEC versus GM-CSF may be greater in earlier-stage disease and treatment-naïve disease, as follows:
    - In patients with stage IIIB and IIIC disease, the DRR was 33% in the T-VEC group and 0% in the GM-CSF group.
    - In patients with stage IV M1a disease, the DRR was 16% in the T-VEC group and 2% in the GM-CSF group.
    - In patients with stage IV M1b disease, the DRR was 3% in the T-VEC group and 4% in the GM-CSF group.
    - In patients with stage IV M1c disease, the DRR was 7% in the T-VEC group and 3% in the GM-CSF group.
    - Patients treated with T-VEC or GM-CSF as first-line therapy had a DRR of 24% versus 0%, respectively. However, patients who received treatment as second-line therapy or greater had a DRR of 10% versus 4%, respectively.
  d. The median duration of exposure to T-VEC was 23 weeks (5.3 months), with 26 patients exposed for more than 1 year. The most common adverse events in the T-VEC group were fatigue (50%), chills (49%), pyrexia (43%), nausea (36%), influenza-like illness (30%), and injection site pain. The rate of discontinuation resulting from toxicity to T-VEC was 4%, versus 2% in the GM-CSF group. Of the ten deaths in patients treated with T-VEC, eight deaths were considered the result of PD-1, salmonella infection, and one myocardial infarction; none were considered related to therapy, based on findings of the investigator.

Precautions: T-VEC is a live attenuated HSV and may cause life-threatening, disseminated herpetic infection. It is contraindicated in immunocompromised or pregnant patients. Health care providers and close contacts should avoid direct contact with injected lesions. Biohazard precautions for preparation, administration, and handling are provided in the label.

Detailed prescribing information by treatment cycle and lesion size are provided in the FDA label (https://www.fda.gov/downloads/BiologicsBloodVaccines/CellularGeneTherapyProducts/ApprovedProducts/UCM469575.pdf?et_cid=36896905&et_rid=1013830964&linkid=http%3a%2f%2fwww.fda.gov%2fdownloads%2fBiologicsBloodVaccines%2fCellularGeneTherapyProducts%2fApprovedProducts%2fUCM469575.pdf).

#### Palliative therapy

Regional lymphadenectomy may be used as palliative care for melanoma that is metastatic to distant, lymph node–bearing areas. Resection may be used as palliative care for isolated metastases to the lung, gastrointestinal tract, bone, or sometimes the brain, with occasional long-term survival.[39-41]

##### Chemotherapy

Dacarbazine was approved in 1970 based on objective response rates. Phase III trials indicate an objective response rate of 10% to 20%, with rare complete responses observed. An impact on OS has not been demonstrated in randomized trials.[6,21,42-44] When used as a control arm for recent registration trials of ipilimumab and vemurafenib in previously untreated patients with metastatic melanoma, dacarbazine was inferior for OS.

Temozolomide, an oral alkylating agent that hydrolyzes to the same active moiety as dacarbazine, appeared to be similar to dacarbazine (IV administration) in a randomized phase III trial with a primary end point of OS. However, the trial was designed for superiority, and the sample size was inadequate to prove equivalency.[43]

The objective response rate to dacarbazine and the nitrosoureas, carmustine and lomustine, is approximately 10% to 20%.[42,45-47] Responses are usually short-lived, ranging from 3 to 6 months, although long-term remissions can occur in a limited number of patients who attain a complete response.[45 ,47]

A randomized trial compared IV dacarbazine with temozolomide, an oral agent. OS was 6.4 months for dacarbazine versus 7.7 months for temozolomide (HR, 1.18; 95% CI, 0.92–1.52). While these data suggested similarity between dacarbazine and temozolomide, no benefit in survival has been demonstrated for either dacarbazine or temozolomide. Therefore, evidence of similarity did not result in FDA approval of temozolomide.[43][Level of evidence A1]

An extended schedule and escalated dose of temozolomide was compared with dacarbazine in a multicenter trial by the European Organisation for Research and Treatment of Cancer (EORTC) (EORTC-18032 [NCT00101218]) that randomly assigned 859 patients. No improvement was seen in OS or PFS for the temozolomide group, and this dose and schedule resulted in more toxicity than standard-dose, single-agent dacarbazine.[48][Level of evidence A1]

Two randomized phase III trials in previously untreated patients with metastatic melanoma (resulting in FDA approval for vemurafenib [21] and ipilimumab [6]) included dacarbazine as the standard therapy arm. Both vemurafenib (in BRAF V600–altered melanoma) and ipilimumab showed superior OS compared with dacarbazine in the two separate trials.

Other agents with modest, single-agent activity include vinca alkaloids, platinum compounds, and taxanes.[45,46]

Attempts to develop combination regimens that incorporate chemotherapy (e.g., multiagent chemotherapy,[49,50] combinations of chemotherapy and tamoxifen,[51-53] and combinations of chemotherapy and immunotherapy [9,10,39-41,49,54]) have not demonstrated an improvement in OS.

A published data meta-analysis of 18 randomized trials (15 of which had survival information) that compared chemotherapy with biochemotherapy (i.e., the same chemotherapy plus interferon alone or with IL-2) reported no impact on OS.[55][Level of evidence A1]

##### Radiation therapy

Although melanoma is a relatively radiation-resistant tumor, palliative radiation therapy may alleviate symptoms. Retrospective studies have shown that symptom relief and some shrinkage of the tumor with radiation therapy may occur in patients with:[56,57]

- Multiple brain metastases.
- Bone metastases.
- Spinal cord compression.

The most effective dose-fractionation schedule for palliation of melanoma metastatic to the bone or spinal cord is unclear, but high-dose-per-fraction schedules are sometimes used to overcome tumor resistance. For more information, visit Cancer Pain.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Robert C, Ribas A, Wolchok JD, et al.: Anti-programmed-death-receptor-1 treatment with pembrolizumab in ipilimumab-refractory advanced melanoma: a randomised dose-comparison cohort of a phase 1 trial. Lancet 384 (9948): 1109-17, 2014.25034862
Robert C, Schachter J, Long GV, et al.: Pembrolizumab versus Ipilimumab in Advanced Melanoma. N Engl J Med 372 (26): 2521-32, 2015.25891173
Schachter J, Ribas A, Long GV, et al.: Pembrolizumab versus ipilimumab for advanced melanoma: final overall survival results of a multicentre, randomised, open-label phase 3 study (KEYNOTE-006). Lancet 390 (10105): 1853-1862, 2017.28822576
Robert C, Long GV, Brady B, et al.: Nivolumab in previously untreated melanoma without BRAF mutation. N Engl J Med 372 (4): 320-30, 2015.25399552
Zhao X, Suryawanshi S, Hruska M, et al.: Assessment of nivolumab benefit-risk profile of a 240-mg flat dose relative to a 3-mg/kg dosing regimen in patients with advanced tumors. Ann Oncol 28 (8): 2002-2008, 2017.28520840
Robert C, Thomas L, Bondarenko I, et al.: Ipilimumab plus dacarbazine for previously untreated metastatic melanoma. N Engl J Med 364 (26): 2517-26, 2011.21639810
Hodi FS, O'Day SJ, McDermott DF, et al.: Improved survival with ipilimumab in patients with metastatic melanoma. N Engl J Med 363 (8): 711-23, 2010.20525992
Yervoy (Ipilimumab): Immune-Mediated Adverse Reaction Management Guide. Princeton, NJ: Bristol-Myers Squibb, 2011. Available online. (https://packageinserts.bms.com/pi/pi_yervoy.pdf)Last accessed May 1, 2025.
Atkins MB, Lotze MT, Dutcher JP, et al.: High-dose recombinant interleukin 2 therapy for patients with metastatic melanoma: analysis of 270 patients treated between 1985 and 1993. J Clin Oncol 17 (7): 2105-16, 1999.10561265 20029994
Atkins MB, Kunkel L, Sznol M, et al.: High-dose recombinant interleukin-2 therapy in patients with metastatic melanoma: long-term survival update. Cancer J Sci Am 6 (Suppl 1): S11-4, 2000.10685652 20148088
Postow MA, Chesney J, Pavlick AC, et al.: Nivolumab and ipilimumab versus ipilimumab in untreated melanoma. N Engl J Med 372 (21): 2006-17, 2015.25891304
Larkin J, Chiarion-Sileni V, Gonzalez R, et al.: Combined Nivolumab and Ipilimumab or Monotherapy in Untreated Melanoma. N Engl J Med 373 (1): 23-34, 2015.26027431
Wolchok JD, Chiarion-Sileni V, Gonzalez R, et al.: Overall Survival with Combined Nivolumab and Ipilimumab in Advanced Melanoma. N Engl J Med 377 (14): 1345-1356, 2017.28889792
Wolchok JD, Chiarion-Sileni V, Rutkowski P, et al.: Final, 10-Year Outcomes with Nivolumab plus Ipilimumab in Advanced Melanoma. N Engl J Med 392 (1): 11-22, 2025.39282897
Tawbi HA, Forsyth PA, Algazi A, et al.: Combined Nivolumab and Ipilimumab in Melanoma Metastatic to the Brain. N Engl J Med 379 (8): 722-730, 2018.30134131
Tawbi HA, Schadendorf D, Lipson EJ, et al.: Relatlimab and Nivolumab versus Nivolumab in Untreated Advanced Melanoma. N Engl J Med 386 (1): 24-34, 2022.34986285
Heidorn SJ, Milagre C, Whittaker S, et al.: Kinase-dead BRAF and oncogenic RAS cooperate to drive tumor progression through CRAF. Cell 140 (2): 209-21, 2010.20141835
Hatzivassiliou G, Song K, Yen I, et al.: RAF inhibitors prime wild-type RAF to activate the MAPK pathway and enhance growth. Nature 464 (7287): 431-5, 2010.20130576
Poulikakos PI, Zhang C, Bollag G, et al.: RAF inhibitors transactivate RAF dimers and ERK signalling in cells with wild-type BRAF. Nature 464 (7287): 427-30, 2010.20179705
Su F, Viros A, Milagre C, et al.: RAS mutations in cutaneous squamous-cell carcinomas in patients treated with BRAF inhibitors. N Engl J Med 366 (3): 207-15, 2012.22256804
Chapman PB, Hauschild A, Robert C, et al.: Improved survival with vemurafenib in melanoma with BRAF V600E mutation. N Engl J Med 364 (26): 2507-16, 2011.21639808
Sosman JA, Kim KB, Schuchter L, et al.: Survival in BRAF V600-mutant advanced melanoma treated with vemurafenib. N Engl J Med 366 (8): 707-14, 2012.22356324
Hauschild A, Grob JJ, Demidov LV, et al.: Dabrafenib in BRAF-mutated metastatic melanoma: a multicentre, open-label, phase 3 randomised controlled trial. Lancet 380 (9839): 358-65, 2012.22735384
Flaherty KT, Robert C, Hersey P, et al.: Improved survival with MEK inhibition in BRAF-mutated melanoma. N Engl J Med 367 (2): 107-14, 2012.22663011
Hodi FS, Friedlander P, Corless CL, et al.: Major response to imatinib mesylate in KIT-mutated melanoma. J Clin Oncol 26 (12): 2046-51, 2008.18421059
Guo J, Si L, Kong Y, et al.: Phase II, open-label, single-arm trial of imatinib mesylate in patients with metastatic melanoma harboring c-Kit mutation or amplification. J Clin Oncol 29 (21): 2904-9, 2011.21690468
Carvajal RD, Antonescu CR, Wolchok JD, et al.: KIT as a therapeutic target in metastatic melanoma. JAMA 305 (22): 2327-34, 2011.21642685
Long GV, Stroyakovskiy D, Gogas H, et al.: Combined BRAF and MEK inhibition versus BRAF inhibition alone in melanoma. N Engl J Med 371 (20): 1877-88, 2014.25265492
Long GV, Stroyakovskiy D, Gogas H, et al.: Dabrafenib and trametinib versus dabrafenib and placebo for Val600 BRAF-mutant melanoma: a multicentre, double-blind, phase 3 randomised controlled trial. Lancet 386 (9992): 444-51, 2015.26037941
Robert C, Karaszewska B, Schachter J, et al.: Improved overall survival in melanoma with combined dabrafenib and trametinib. N Engl J Med 372 (1): 30-9, 2015.25399551
Robert C, Grob JJ, Stroyakovskiy D, et al.: Five-Year Outcomes with Dabrafenib plus Trametinib in Metastatic Melanoma. N Engl J Med 381 (7): 626-636, 2019.31166680
Larkin J, Ascierto PA, Dréno B, et al.: Combined vemurafenib and cobimetinib in BRAF-mutated melanoma. N Engl J Med 371 (20): 1867-76, 2014.25265494
Dummer R, Ascierto PA, Gogas HJ, et al.: Encorafenib plus binimetinib versus vemurafenib or encorafenib in patients with BRAF-mutant melanoma (COLUMBUS): a multicentre, open-label, randomised phase 3 trial. Lancet Oncol 19 (5): 603-615, 2018.29573941
Dummer R, Ascierto PA, Gogas HJ, et al.: Overall survival in patients with BRAF-mutant melanoma receiving encorafenib plus binimetinib versus vemurafenib or encorafenib (COLUMBUS): a multicentre, open-label, randomised, phase 3 trial. Lancet Oncol 19 (10): 1315-1327, 2018.30219628
Gutzmer R, Stroyakovskiy D, Gogas H, et al.: Atezolizumab, vemurafenib, and cobimetinib as first-line treatment for unresectable advanced BRAFV600 mutation-positive melanoma (IMspire150): primary analysis of the randomised, double-blind, placebo-controlled, phase 3 trial. Lancet 395 (10240): 1835-1844, 2020.32534646
Chesney J, Lewis KD, Kluger H, et al.: Efficacy and safety of lifileucel, a one-time autologous tumor-infiltrating lymphocyte (TIL) cell therapy, in patients with advanced melanoma after progression on immune checkpoint inhibitors and targeted therapies: pooled analysis of consecutive cohorts of the C-144-01 study. J Immunother Cancer 10 (12): , 2022.36600653
Medina T, Chesney JA, Whitman E, et al.: Long-term efficacy and safety of lifileucel tumor-infiltrating lymphocyte (TIL) cell therapy in patients with advanced melanoma: a 4-year analysis of the C-144–01 study. [Abstract] J Immunother Cancer 11 (Suppl 1): A-776, 873, 2023.
Andtbacka RH, Kaufman HL, Collichio F, et al.: Talimogene Laherparepvec Improves Durable Response Rate in Patients With Advanced Melanoma. J Clin Oncol 33 (25): 2780-8, 2015.26014293
Leo F, Cagini L, Rocmans P, et al.: Lung metastases from melanoma: when is surgical treatment warranted? Br J Cancer 83 (5): 569-72, 2000.10944593 20403919
Ollila DW, Hsueh EC, Stern SL, et al.: Metastasectomy for recurrent stage IV melanoma. J Surg Oncol 71 (4): 209-13, 1999.10440757 99370120
Gutman H, Hess KR, Kokotsakis JA, et al.: Surgery for abdominal metastases of cutaneous melanoma. World J Surg 25 (6): 750-8, 2001.11376411 21270604
Chapman PB, Einhorn LH, Meyers ML, et al.: Phase III multicenter randomized trial of the Dartmouth regimen versus dacarbazine in patients with metastatic melanoma. J Clin Oncol 17 (9): 2745-51, 1999.10561349 20030078
Middleton MR, Grob JJ, Aaronson N, et al.: Randomized phase III study of temozolomide versus dacarbazine in the treatment of patients with advanced metastatic malignant melanoma. J Clin Oncol 18 (1): 158-66, 2000.10623706
Avril MF, Aamdal S, Grob JJ, et al.: Fotemustine compared with dacarbazine in patients with disseminated malignant melanoma: a phase III study. J Clin Oncol 22 (6): 1118-25, 2004.15020614
Anderson CM, Buzaid AC, Legha SS: Systemic treatments for advanced cutaneous melanoma. Oncology (Huntingt) 9 (11): 1149-58; discussion 1163-4, 1167-8, 1995.8703684 96267655
Wagner JD, Gordon MS, Chuang TY, et al.: Current therapy of cutaneous melanoma. Plast Reconstr Surg 105 (5): 1774-99; quiz 1800-1, 2000.10809113 20267110
Mays SR, Nelson BR: Current therapy of cutaneous melanoma. Cutis 63 (5): 293-8, 1999.10349545 99279162
Patel PM, Suciu S, Mortier L, et al.: Extended schedule, escalated dose temozolomide versus dacarbazine in stage IV melanoma: final results of a randomised phase III study (EORTC 18032). Eur J Cancer 47 (10): 1476-83, 2011.21600759
Kirkwood JM, Strawderman MH, Ernstoff MS, et al.: Interferon alfa-2b adjuvant therapy of high-risk resected cutaneous melanoma: the Eastern Cooperative Oncology Group Trial EST 1684. J Clin Oncol 14 (1): 7-17, 1996.8558223 96140275
Kirkwood JM, Ibrahim JG, Sondak VK, et al.: High- and low-dose interferon alfa-2b in high-risk melanoma: first analysis of intergroup trial E1690/S9111/C9190. J Clin Oncol 18 (12): 2444-58, 2000.10856105 20314663
Kirkwood JM, Ibrahim J, Lawson DH, et al.: High-dose interferon alfa-2b does not diminish antibody response to GM2 vaccination in patients with resected melanoma: results of the Multicenter Eastern Cooperative Oncology Group Phase II Trial E2696. J Clin Oncol 19 (5): 1430-6, 2001.11230488 21142874
Hancock BW, Wheatley K, Harris S, et al.: Adjuvant interferon in high-risk melanoma: the AIM HIGH Study--United Kingdom Coordinating Committee on Cancer Research randomized study of adjuvant low-dose extended-duration interferon Alfa-2a in high-risk resected malignant melanoma. J Clin Oncol 22 (1): 53-61, 2004.14665609
Koops HS, Vaglini M, Suciu S, et al.: Prophylactic isolated limb perfusion for localized, high-risk limb melanoma: results of a multicenter randomized phase III trial. European Organization for Research and Treatment of Cancer Malignant Melanoma Cooperative Group Protocol 18832, the World Health Organization Melanoma Program Trial 15, and the North American Perfusion Group Southwest Oncology Group-8593. J Clin Oncol 16 (9): 2906-12, 1998.9738557 98408937
Lee ML, Tomsu K, Von Eschen KB: Duration of survival for disseminated malignant melanoma: results of a meta-analysis. Melanoma Res 10 (1): 81-92, 2000.10711644 20174786
Ives NJ, Stowe RL, Lorigan P, et al.: Chemotherapy compared with biochemotherapy for the treatment of metastatic melanoma: a meta-analysis of 18 trials involving 2,621 patients. J Clin Oncol 25 (34): 5426-34, 2007.18048825
Rate WR, Solin LJ, Turrisi AT: Palliative radiotherapy for metastatic malignant melanoma: brain metastases, bone metastases, and spinal cord compression. Int J Radiat Oncol Biol Phys 15 (4): 859-64, 1988.2460420 89033200
Herbert SH, Solin LJ, Rate WR, et al.: The effect of palliative radiation therapy on epidural compression due to metastatic malignant melanoma. Cancer 67 (10): 2472-6, 1991.1707746 91199011

## Latest Updates to This Summary (05/02/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Treatment of Stage II Melanoma

Revised text about the results of a trial that randomly assigned patients with completely resected stage IIB or stage IIC melanoma to receive either pembrolizumab or placebo (cited Luke et al. as reference 19).

Treatment of Resectable Stage III Melanoma

Revised text about the final analysis results of a multinational double-blind trial that randomly assigned patients with stage IIIA, IIIB, or IIIC melanoma with BRAF V600E or V600K pathogenic variants who underwent completion lymphadenectomy to receive either dabrafenib plus trametinib or two matched placebo tablets (cited Long et al. as reference 32).

Treatment of Unresectable Stage III, Stage IV, and Recurrent Melanoma

Revised the list of treatment options for unresectable stage III, stage IV, and recurrent melanoma to include tumor-infiltrating lymphocyte therapy.

Revised text about the final analysis results of an international double-blind trial that randomly assigned 945 previously untreated patients with unresectable stage III or IV melanoma to receive nivolumab plus placebo, nivolumab plus ipilimumab followed by nivolumab, or ipilimumab plus placebo (cited Wolchok et al. as reference 14).

Added Tumor-infiltrating lymphocyte therapy as a new subsection.

This summary is written and maintained by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of melanoma. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewer for Melanoma Treatment is:

- Shaheer A. Khan, PhD (Columbia University Irving Medical Center)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Adult Treatment Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Adult Treatment Editorial Board. PDQ Melanoma Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/skin/hp/melanoma-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389469]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).